# Childhood Soft Tissue Sarcoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood soft tissue sarcoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Childhood Soft Tissue Sarcoma

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[1-3] Childhood and adolescent cancer survivors require close monitoring because cancer therapy side effects may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Pediatric soft tissue sarcomas are a heterogenous group of malignant tumors that originate from primitive mesenchymal tissue and account for 6% of all childhood tumors (rhabdomyosarcomas, 3%; other soft tissue sarcomas, 3%).[2] For more information, see the Histopathological Classification of Childhood Soft Tissue Sarcoma section.

Rhabdomyosarcoma, a tumor of striated muscle, is the most common soft tissue sarcoma in children. It accounts for 50% of the soft tissue sarcomas in children aged 0 to 14 years.[2] For more information, see Childhood Rhabdomyosarcoma Treatment.

In pediatrics, the remaining soft tissue sarcomas are commonly referred to as nonrhabdomyosarcomatous soft tissue sarcomas (NRSTS) and account for approximately 3.5% of all childhood tumors.[2,4] This summary discusses the treatment of NRSTS.

NRSTS are often classified according to the normal tissue types from which they are derived. These types include various connective tissues, peripheral nervous system tissue, smooth muscle tissue, and vascular tissue. The classification also includes undifferentiated tumors that are not clearly related to specific tissue types. For more information about vascular tumors in children, see Childhood Vascular Tumors Treatment.

### Incidence of Soft Tissue Sarcoma by Age and Histology

The distribution of soft tissue sarcomas by histology and age, based on the Surveillance, Epidemiology, and End Results (SEER) Program information from 2000 to 2015, is depicted in Table 1. The distribution of histological subtypes by age is also shown in Figure 2.

Table 1. Age Distribution of Soft Tissue Sarcomas in Children Aged 0 to 19 Years (SEER 2000–2015)^a^

| | Age <5 y | Age 5–9 y | Age 10–14 y | Age 15–19 y | Age <20 y | All Ages (Including Adults)
All soft tissue and other extraosseous sarcomas | | 1,124 | 773 | 1,201 | 1,558 | 4,656 | 80,269
Rhabdomyosarcomas | | 668 | 417 | 382 | 327 | 1,794 | 3,284
Fibrosarcomas, peripheral nerve, and other fibrous neoplasms | | 137 | 64 | 112 | 181 | 494 | 6,645
| Fibroblastic and myofibroblastic tumors | 114 | 33 | 41 | 77 | 265 | | 4,228
| Nerve sheath tumors | 23 | 31 | 70 | 102 | 226 | | 2,303
| Other fibromatous neoplasms | 0 | 0 | 1 | 2 | 3 | | 114
Kaposi sarcoma | | 2 | 1 | 2 | 10 | 15 | 7,722
Other specified soft tissue sarcomas | | 237 | 238 | 559 | 865 | 1,899 | 49,004
| Ewing tumor and Askin tumor of soft tissue | 37 | 36 | 72 | 113 | 258 | | 596
| pPNET of soft tissue | 24 | 23 | 42 | 56 | 145 | | 402
| Extrarenal rhabdoid tumor | 75 | 8 | 9 | 4 | 96 | | 205
| Liposarcomas | 4 | 6 | 37 | 79 | 126 | | 10,749
| Fibrohistiocytic tumors | 43 | 73 | 142 | 223 | 481 | | 13,531
| Leiomyosarcomas | 11 | 14 | 19 | 41 | 85 | | 14,107
| Synovial sarcomas | 12 | 39 | 141 | 210 | 402 | | 2,608
| Blood vessel tumors | 12 | 9 | 11 | 32 | 64 | | 4,238
| Osseous and chondromatous neoplasms of soft tissue | 1 | 6 | 16 | 14 | 37 | | 1,018
| Alveolar soft parts sarcoma | 4 | 5 | 22 | 33 | 64 | | 211
| Miscellaneous soft tissue sarcomas | 14 | 19 | 48 | 60 | 141 | | 1,339
Unspecified soft tissue sarcomas | | 80 | 53 | 146 | 175 | 454 | 13,614

pPNET = peripheral primitive neuroectodermal tumors; SEER = Surveillance, Epidemiology, and End Results.

^a^Source: SEER database.[5]

Soft tissue sarcomas include both rhabdomyosarcomas and NRSTS. NRSTS are more common in adolescents and adults.[6] Most of the information regarding treatment and natural history of the disease in younger patients has been based on studies in adult patients. The distributions of soft tissue sarcomas by age according to stage (Figure 1), histological subtype (Figure 2), and tumor site (Figure 3) are shown below.[7]

Figure 1. The distribution of soft tissue sarcomas by age according to stage.

Chart showing the distribution of nonrhabdomyosarcomatous soft tissue sarcomas by age according to stage.

Figure 2. The distribution of soft tissue sarcomas by age according to histological subtype.

Chart showing the distribution of nonrhabdomyosarcomatous soft tissue sarcomas by age according to histologic subtype.

Figure 3. The distribution of soft tissue sarcomas by age according to tumor site.

Chart showing the distribution of nonrhabdomyosarcomatous soft tissue sarcomas by age according to tumor site.

### Risk Factors

Some genetic factors and external exposures have been associated with the development of NRSTS, including the following:

- Genetic factors:
  - Li-Fraumeni syndrome: Patients with Li-Fraumeni syndrome (usually resulting from heritable cancer-associated changes of the TP53 tumor suppressor gene) have an increased risk of developing soft tissue tumors (mostly NRSTS), bone sarcomas, breast cancer, brain tumors, and acute leukemia.[8,9]
  - Familial adenomatous polyposis: Patients with familial adenomatous polyposis are at increased risk of developing desmoid-type fibromatosis.[10]
  - RB1 gene: Germline pathogenic variants of the RB1 gene have been associated with an increased risk of developing soft tissue sarcoma, particularly leiomyosarcoma, and the risk appears higher among those younger than 1 year who were treated with alkylating agents.[11,12]
  - SMARCB1 gene: Germline pathogenic variants or deletions of the SMARCB1 gene are associated with an increased risk of developing extrarenal rhabdoid tumors.[13] For more information about SMARCB1 and rhabdoid tumor predisposition syndrome type 1, see Rhabdoid Tumor Predisposition Syndrome Type 1.
  - Neurofibromatosis type 1: Approximately 4% of patients with neurofibromatosis type 1 develop malignant peripheral nerve sheath tumors, which usually develop after a long latency. Some patients develop multiple lesions.[14-16]
  - Werner syndrome: Werner syndrome is characterized by spontaneous chromosomal instability, resulting in increased susceptibility to cancer and premature aging. An excess of soft tissue sarcomas has been reported in patients with Werner syndrome.[17]
  - Tuberous sclerosis complex: Tuberous sclerosis complex is associated with the development of various tumors showing perivascular epithelioid cell differentiation (PEComas), including lymphangioleiomyomatosis and hepatic and renal angiomyolipomas.[18-20]
  - Adenosine deaminase–deficient severe combined immunodeficiency: Patients with adenosine deaminase–deficient severe combined immunodeficiency are at increased risk of developing multicentric dermatofibrosarcoma protuberans, which usually presents at an average age of 8.9 years.[21]
- External exposures:
  - Radiation: Some NRSTS (particularly malignant fibrous histiocytoma) can develop within a previously irradiated site.[22-26]
  - Epstein-Barr virus (EBV) infection in patients with AIDS: Some NRSTS (e.g., leiomyosarcoma) have been linked to EBV infection in patients with AIDS.[22,27]

### Clinical Presentation

NRSTS can develop in any part of the body, but they arise most commonly in the trunk and extremities.[28-30] Although rare, these tumors can arise in brain tissue and are treated according to the histological type.[31]

NRSTS can present initially as an asymptomatic solid mass, or they may be symptomatic because of local invasion or impact on adjacent anatomical structures. Systemic symptoms (e.g., fever, weight loss, and night sweats) are rare. Hypoglycemia and hypophosphatemic rickets have been reported in cases of hemangiopericytoma, which was identified as a solitary fibrous tumor and is now included within myofibroma in the revised World Health Organization (WHO) classification. Hyperglycemia has been noted in patients with fibrosarcoma of the lung.[32]

### Diagnostic and Staging Evaluation

When a suspicious lesion is identified, it is crucial to perform a complete workup, followed by adequate biopsy. The lesion is imaged before initiating any intervention using the following procedures:

- Plain films. Plain films can be used to rule out bone involvement and detect calcifications that may be seen in soft tissue tumors such as extraskeletal osteosarcoma or synovial sarcoma.
- Computed tomography (CT). Chest CT is essential to assess the presence of metastases. An abdominal CT can be used to image intra-abdominal tumors, such as liposarcoma. Patients with NRSTS who were treated in 11 centers as part of the European paediatric Soft Tissue Sarcoma Study Group (EpSSG) were retrospectively assessed to evaluate the impact of indeterminate pulmonary nodules identified on chest CT.[33] Of the 206 patients examined, 109 (52.9%) did not have any nodules, 78 (38%) had at least one indeterminate nodule, and 19 (9.2%) had nodules meeting the definition of metastases. The 5-year event-free survival (EFS) rate was 78.5% (95% confidence interval [CI], 69.4%–85.1%) for patients without nodules and 69.6% (95% CI, 57.9%–78.7%) for patients with indeterminate nodules (P = .135). The 5-year overall survival (OS) rate was 87.4% (95% CI, 79.3%–92.5%) for patients without nodules and 79.0% (95% CI, 67.5%–86.8%) for patients with indeterminate nodules (P = .086).
- Magnetic resonance imaging (MRI). MRI may be essential for a surgeon to achieve adequate surgical margins. MRI can be used to image intra-abdominal tumors, such as liposarcoma, and is essential for extremity lesions.
- Positron emission tomography (PET) scan and bone scan. In a retrospective study, 46 PET scans were completed in 25 pediatric patients with soft tissue sarcoma.[34] The positive predictive value of finding metastatic disease was 89%, and the negative predictive value was 67%. A small retrospective study of nine patients with NRSTS suggested that PET-CT was more accurate and cost-effective than either modality alone in identifying distant metastatic disease.[35] The use of this modality in pediatric NRSTS has not been studied prospectively.

The imaging characteristics of some tumors can be highly suggestive of that particular diagnosis. For example, the imaging characteristics of pediatric low-grade fibromyxoid sarcoma and alveolar soft part sarcoma have been described and can aid in the diagnosis of these rare neoplasms.[36]

#### Biopsy strategies

Although NRSTS are pathologically distinct from rhabdomyosarcoma and Ewing sarcoma, the classification of childhood NRSTS type is often difficult. Core-needle biopsy, incisional biopsy, or excisional biopsy can be used to diagnose NRSTS. If possible, the surgeon who will perform the definitive resection needs to be involved in the biopsy decision. Poorly placed incisional or needle biopsies may adversely affect the ability to achieve negative margins.

Needle biopsy techniques must ensure adequate tissue sampling. Given the diagnostic importance of translocations and other molecular changes, a core-needle biopsy or small incisional biopsy that obtains adequate tumor tissue is crucial to allow for conventional histological and immunocytochemical analysis and other studies such as light and electron microscopy, cytogenetics, fluorescence in situ hybridization, and molecular pathology.[37,38]

The acquisition of multiple cores of tissue may be required. Of 530 suspected soft tissue masses in (largely adult) patients who underwent core-needle biopsies, 426 (80%) were proven to be soft tissue tumors, 225 (52.8%) of which were malignant. Core-needle biopsy was able to differentiate soft tissue sarcomas from benign lesions with a sensitivity of 96.3% and a specificity of 99.4%. Tumor subtype was accurately assigned in 89.5% of benign lesions and in 88% of soft tissue sarcomas. The biopsy complication rate was 0.4%.[39]

Considerations related to a biopsy procedure are as follows:

- Core-needle biopsy for a deep-seated tumor can lead to formation of a hematoma, which affects subsequent resection and/or radiation (because the hematoma should be covered in the irradiated volume).
- Fine-needle biopsy is usually not recommended because it is difficult to determine the accurate histological diagnosis and grade of the tumor in this heterogeneous group of tumors.
- Image guidance using ultrasonography, CT scan, or MRI may be necessary to ensure a representative biopsy.[40] Image guidance is particularly helpful in deep lesions and to avoid cystic changes or necrotic tumors.[41]
- Incisional biopsies must not compromise subsequent wide local excision.
- Excisional biopsy of the lesion is only appropriate for small superficial lesions (<3 cm in size) and are discouraged.[42,43] If an excisional biopsy is contemplated, then MRI of the area is recommended to define the area of involvement as subsequent surgery or radiation therapy may be needed.
- Various institutional series have demonstrated the feasibility and effectiveness of sentinel lymph node biopsy as a staging procedure in pediatric patients with soft tissue sarcomas.[44-49] The utility of sentinel node biopsy is currently limited to epithelioid sarcoma, clear cell sarcoma, and rhabdomyosarcoma of the trunk and extremities.[50]
  In a prospective study of pediatric patients with sarcoma who underwent sentinel lymph node biopsy, 28 patients were examined. Sentinel lymph node biopsy was positive in 7 of the 28 patients, including 3 patients (43%) who had negative PET-CT scans. PET-CT overestimated and suggested nodal involvement in 14 patients, more than what was confirmed by sentinel lymph node biopsy. The findings from the sentinel lymph node biopsies resulted in altering therapy for all seven patients who were determined to have metastatic disease. As indicated by previous reports, epithelioid sarcoma and clear cell sarcoma were the two NRSTS included in this study.[50]
- In the ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) study, patients with epithelioid sarcoma, clear cell sarcoma, or radiographically enlarged nodes underwent regional node sampling. Nodal metastases were identified in 20 patients (3.8%), and all but one of these patients had radiographic evidence of nodal involvement. The most common histologies included epithelioid sarcoma (18%), angiosarcoma (17%), and clear cell sarcoma (14%). Patients with isolated nodal metastases had a similar outcome to those who did not have distant metastases (5-year OS rates, 85% vs. 87%). Sentinel lymph node biopsies were encouraged but not required for this study. A sentinel lymph node biopsy was not done in most patients because they had clinically enlarged nodes. Of note, three patients without clinical evidence of lymph node metastasis at study entry experienced lymph node basin failure. One of these patients had three lymph nodes in two different lymph node basins sampled by sentinel lymph node biopsy that were pathologically negative.[51]
  Transverse extremity incisions are avoided to reduce skin loss at re-excision and because they require a greater cross-sectional volume of tissue to be covered in the radiation field. Other extensive surgical procedures are also avoided before definitive diagnosis.

For these reasons, open biopsy or multiple core-needle biopsies are strongly encouraged so that adequate tumor tissue can be obtained to allow crucial studies to be performed and to avoid limiting future treatment options.

#### Unplanned resection

In children with unplanned resection of NRSTS, primary re-excision is frequently recommended because many patients will have tumor present in the re-excision specimen.[52,53] A single-institution analysis of adolescents and adults compared patients who had unplanned excisions of soft tissue sarcoma to stage-matched controls. In this retrospective analysis, unplanned initial excision of soft tissue sarcoma resulted in increased risk of local recurrence, metastasis, and death. This increased risk was greatest for high-grade tumors.[54][Level of evidence C1] In this case, a second resection is expected.

#### Chromosomal abnormalities

Many NRSTS are characterized by chromosomal abnormalities. Some of these chromosomal translocations lead to a fusion of two disparate genes. The resulting fusion transcript can be readily detected by using polymerase chain reaction–based techniques, thus facilitating the diagnosis of those neoplasms that have translocations.

Some of the most frequent aberrations seen in NRSTS are listed in Table 2.

Table 2. Frequent Chromosomal Aberrations Seen in Nonrhabdomyosarcomatous Soft Tissue Sarcoma^a^

Histology | Chromosomal Aberrations | Genes Involved
Alveolar soft part sarcoma | t(x;17)(p11.2;q25) | ASPSCR1::TFE3 [60-62]
Angiomatoid fibrous histiocytoma | t(12;16)(q13;p11), t(2;22)(q33;q12), t(12;22)(q13;q12) | FUS::ATF1, EWSR1::CREB1,[63] EWSR1::ATF1
BCOR-rearranged sarcomas | inv(X)(p11.4;p11.2) | BCOR::CCNB3
CIC-rearranged sarcomas | t(4;19)(q35;q13), t(10;19)(q26;q13) | CIC::DUX4
Clear cell sarcoma | t(12;22)(q13;q12), t(2;22)(q33;q12) | EWSR1::ATF1, EWSR1::CREB1 [64]
Congenital (infantile) fibrosarcoma/mesoblastic nephroma | t(12;15)(p13;q25) | ETV6::NTRK3
Dermatofibrosarcoma protuberans | t(17;22)(q22;q13) | COL1A1::PDGFB
Desmoid fibromatosis | Trisomy 8 or 20, loss of 5q21 | CTNNB1 or APC variants
Desmoplastic small round cell tumors | t(11;22)(p13;q12) | EWSR1::WT1 [65,66]
Epithelioid hemangioendothelioma | t(1;3)(p36;q25) [67] | WWTR1::CAMTA1
Epithelioid sarcoma | Inactivation of SMARCB1 | SMARCB1
Extraskeletal myxoid chondrosarcoma | t(9;22)(q22;q12), t(9;17)(q22;q11), t(9;15)(q22;q21), t(3;9)(q11;q22) | EWSR1::NR4A3, TAF2N::NR4A3, TCF12::NR4A3, TFG::NR4A3
Hemangiopericytoma (myofibroma) | t(12;19)(q13;q13.3) and t(13;22)(q22;q13.3) | LMNA::NTRK1 [68]
Infantile fibrosarcoma | t(12;15)(p13;q25) | ETV6::NTRK3
Inflammatory myofibroblastic tumor | t(1;2)(q23;q23), t(2;19)(q23;q13), t(2;17)(q23;q23), t(2;2)(p23;q13), t(2;11)(p23;p15) [69] | TPM3::ALK, TPM4::ALK, CLTC::ALK, RANBP2::ALK, CARS1::ALK, RAS, ROS1 [70,71]
Infantile myofibromatosis | Gain-of-function variants | PDGFRB [72]
Low-grade fibromyxoid sarcoma | t(7;16)(q33;p11), t(11;16)(p11;p11) | FUS::CREB3L2, FUS::CREB3L1
Malignant peripheral nerve sheath tumor | 17q11.2, loss or rearrangement of 10p, 11q, 17q, 22q | NF1
Mesenchymal chondrosarcoma | Del(8)(q13.3q21.1) | HEY1::NCOA2
Myoepithelioma | t(19;22)(q13;q12), t(1;22)(q23;q12), t(6;22)(p21;q12) | EWSR1::ZNF44, EWSR1::PBX1, EWSR1::POU5F1
Myxoid/round cell liposarcoma | t(12;16)(q13;p11), t(12;22)(q13;q12) | FUS::DDIT3, EWSR1::DDIT3
Primitive myxoid mesenchymal tumor of infancy | Internal tandem duplication | BCOR
Rhabdoid tumor | Inactivation of SMARCB1 | SMARCB1
Sclerosing epithelioid fibrosarcoma | t(11;22)(p11;q12), t(19;22)(p13;q12) | EWSR1::CREB3L1, EWSR1::CREB3L3
Solitary fibrous tumor | inv(12)(q13q13) | NAB2::STAT6
Synovial sarcoma | t(x;18)(p11.2;q11.2) | SS18::SSX
Tenosynovial giant cell tumor | t(1;2)(p13;q35) | COL6A3::CSF1

^a^Adapted from Sandberg,[55] Slater et al.,[56] Mertens et al.,[57] Romeo,[58] and Schaefer et al.[59]

### Prognosis and Prognostic Factors

The prognosis of NRSTS varies greatly depending on the following factors:[73-75]

- Site of the primary tumor.
- Tumor size.
- Tumor grade. For more information, see the Soft Tissue Sarcoma Tumor Pathological Grading System section.
- Tumor histology.
- Depth of tumor invasion.
- Presence of metastases and site of the metastatic tumor.
- Resectability of the tumor.
- Use of radiation therapy.

In a review of a large adult series of NRSTS, patients with superficial extremity sarcomas had a better prognosis than did patients with deep tumors. This may be a reflection of differences in resectability. Thus, in addition to grade and size, the depth of invasion of the tumor should be considered.[76]

Data specific to NRSTS in children and adolescents are difficult to separate. Several adult and pediatric series have shown that patients with large or invasive tumors have a significantly worse prognosis than do those with small, noninvasive tumors. A retrospective review of soft tissue sarcomas (rhabdomyosarcoma and NRSTS) in children and adolescents suggests that the 5-cm cutoff used for adults with soft tissue sarcoma may not be ideal for smaller children, especially infants. The review identified an interaction between tumor diameter and body surface area.[77] This relationship has been questioned in a rhabdomyosarcoma study and requires further study to determine the therapeutic implications of the observation.[78]

Some pediatric NRSTS are associated with a better outcome. For instance, patients with infantile fibrosarcoma who present at age 4 years or younger have an excellent prognosis. This excellent outcome occurs because surgery alone can cure a significant number of these patients and infantile fibrosarcoma is highly chemosensitive. This tumor also responds well to larotrectinib, a specific tropomyosin receptor kinase inhibitor.[22,79]

#### Prognosis based on the Children's Oncology Group (COG) ARST0332 trial

Soft tissue sarcomas in older children and adolescents often behave similarly to those in adult patients.[22,80] A large, prospective, multinational COG study (ARST0332 [NCT00346164] (https://www.cancer.gov/clinicaltrials/NCT00346164)) enrolled newly diagnosed patients younger than 30 years. Patients were assigned to treatment based on their risk group. Risk groups were defined by the presence of metastasis, tumor resectability and margins, and tumor size and grade. For more information, see Figure 4.[81][Level of evidence B4]

Figure 4. Risk group and treatment assignment for the Children’s Oncology Group ARST0332 trial. Reprinted from The Lancet Oncology, Volume 21 (Issue 1), Spunt SL, Million L, Chi YY, et al., A risk-based treatment strategy for non-rhabdomyosarcoma soft-tissue sarcomas in patients younger than 30 years (ARST0332): a Children's Oncology Group prospective study, Pages 145–161, Copyright © 2020, with permission from Elsevier.

Diagram showing risk group and treatment assignment for the Children’s Oncology Group ARST0332 trial.

Each patient was assigned to one of three risk groups and one of four treatment groups. The risk groups were as follows:[81]

1. Low risk: Nonmetastatic R0 (resection was complete with negative microscopic margins) or R1 (microscopically positive margins) low-grade tumor, or ≤5 cm R1 high-grade tumor.
2. Intermediate risk: Nonmetastatic R0 or R1 >5 cm high-grade tumor, or unresected tumor of any size or grade.
3. High risk: Metastatic tumor.

The treatment groups were as follows:

1. Surgery alone (n = 205).
2. Radiation therapy (55.8 Gy) (n = 17).
3. Chemoradiation therapy (chemotherapy and 55.8 Gy radiation therapy) (n = 111).
4. Neoadjuvant chemoradiation therapy (chemotherapy and 45 Gy radiation therapy, then surgery and radiation therapy boost based on margins with continued chemotherapy) (n = 196).

Chemotherapy included six cycles of ifosfamide (3 g/m^2^ per dose) given intravenously on days 1 through 3 and five cycles of doxorubicin (37.5 mg/m^2^ per dose) given intravenously on days 1 to 2 every 3 weeks, with the sequence adjusted based on the timing of surgery or radiation therapy.

For the 550 patients enrolled, 529 evaluable patients were included in the analysis. At a median follow-up of 6.5 years (interquartile range [IQR], 4.9–7.9), the survival results are shown in Table 3.

Table 3. Survival Results for the Children's Oncology Group ARST0332 Trial

| 5-Year Event-Free Survival | | 5-Year Overall Survival
Risk Group | Events/Patients | Estimate, % (95% CI) | Events/Patients | Estimate, % (95% CI)
Low | 26/222 | 88.9 (84.0–93.8) | 10/222 | 96.2 (93.2–99.2)
Intermediate | 84/227 | 65.0 (58.2–71.8) | 55/227 | 79.2 (73.4–85.0)
High | 63/80 | 21.2 (11.4–31.1) | 52/80 | 35.5 (23.6–47.4)
Surgical Margin
R0 | 44/252 | 83.6 (78.3–89.0) | 22/252 | 92.8 (89.1–96.5)
R1 | 29/81 | 66.2 (54.8–77.5) | 17/81 | 79.7 (70.0–89.5)
R2 | 100/196 | 49.2 (41.4–57.0) | 78/196 | 62.7 (55.2–70.3)

CI = confidence interval; R0 = completely excised with negative microscopic margins; R1 = grossly excised but with positive microscopic margins; R2 = less than complete gross excision.

The COG ARST0332 trial was a risk-based stratification study. Overall, local control after radiation therapy was as follows: R0, 106 of 109 patients (97%); R1, 51 of 60 patients (85%); and R2/unresectable, 2 of 6 patients (33%). Local recurrence predictors included extent of delayed resection (P < .001), imaging response before delayed surgery (P < .001), histological subtype (P < .001), and no radiation therapy (P = .046). The 5-year EFS was significantly lower for patients unable to undergo R0 or R1 resection (P = .0003).[82]

Pediatric patients with unresected localized NRSTS have a poor outcome. Only about one-third of patients treated with multimodality therapy remain disease free.[73,83]; [84,85][Level of evidence C1] In an Italian review of 30 patients with NRSTS at visceral sites, only ten patients survived at 5 years. Unfavorable prognostic factors included inability to achieve complete resection, large tumor size, tumor invasion, histological subtype, and lung-pleura sites.[86][Level of evidence C1]

#### Prognosis based on the European paediatric Soft Tissue Sarcoma Study Group (EpSSG) NRSTS 2005 study

The EpSSG conducted a prospective trial for patients younger than 21 years with NRSTS. They reported an analysis of 206 patients with synovial sarcoma and 363 with adult-type NRSTS. Patients were treated according to assigned risk groups. For more information, see Figure 5.[87] With a median follow-up of 80 months (interquartile range, 54.3–111.3) for the 467 surviving patients, the 5-year EFS rate was 73.7% (95% CI, 69.7%–77.2%), and the OS rate was 83.8% (95% CI, 80.3%–86.7%). The survival by treatment groups are shown in Table 4.[87]

Figure 5. Treatment plan for patients with synovial sarcoma (https://www.sciencedirect.com/topics/medicine-and-dentistry/synovial-sarcoma) or adult-type non-rhabdomyosarcoma soft tissue sarcomas (https://www.sciencedirect.com/topics/medicine-and-dentistry/soft-tissue-sarcoma). Patients were divided into four treatment groups based on surgical stage, tumour size, nodal involvement, tumour grade (according to the Fédération Nationale des Centres de Lutte Contre le Cancer grading system for adult-type non-rhabdomyosarcoma soft tissue sarcomas), and tumour site (for synovial sarcoma). I+D = ifosfamide (3.0 g/m^2^ per day intravenously for 3 days) plus doxorubicin (37.5 mg/m^2^ per day intravenously for 2 days). I = ifosfamide (3.0 g/m^2^ per day intravenously for 2 days). IRS = Intergroup Rhabdomyosarcoma Study. N1 = nodal involvement. S = delayed surgery. Reprinted from The Lancet Child & Adolescent Health (https://www.sciencedirect.com/journal/the-lancet-child-and-adolescent-health), Volume 5, Issue 8, Ferrari A, van Noesel MM, Brennan B, et al., Paediatric non-rhabdomyosarcoma soft tissue sarcomas: the prospective NRSTS 2005 study by the European paediatric Soft Tissue Sarcoma Study Group (EpSSG), Pages 546-558, Copyright 2021, with permission from Elsevier.

Figure showing a treatment plan for patients with synovial sarcoma or adult-type non-rhabdomyosarcoma soft tissue sarcomas.

Table 4. Survival Outcomes by Treatment Groups in the EpSSG NRSTS 2005 Study

Treatment Group | 5-Year Event-Free Survival Rate (95% CI) | 5-Year Overall Survival Rate (95% CI) | Local Recurrence Rate
Surgery alone | 91.4% (87.0%–94.4%) | 98.1% (95.0%–99.3%) | 7.6% (19/250)
Adjuvant radiation therapy alone (n = 17) | 75.5% (46.9%–90.1%) | 88.2% (60.6%–96.9%) | 6.7% (1/15)
Adjuvant chemotherapy ± radiation therapy (n = 93) | 65.6% (54.8%–74.5%) | 75.8% (65.3%–83.5%) | 10.8% (7/65)
Neoadjuvant chemotherapy ± radiation therapy (n = 209) | 56.4% (49.3%–63.0%) | 70.4% (63.3%–76.4%) | 14.2% (16/113)

CI = confidence interval; EpSSG = European paediatric Soft Tissue Sarcoma Study Group; NRSTS = nonrhabdomyosarcomatous soft tissue sarcomas.

Treatment failures specifically for the neoadjuvant therapy treatment groups are shown in Table 5.[87]

Table 5. Treatment Failures for Specific Neoadjuvant Therapy Groups in the EpSSG NRSTS 2005 Study^a^

Treatment | Local Failure (No. of Patients) | Local + Metastatic Failure (No. of Patients) | Metastatic Failure (No. of Patients)
Radiation therapy alone (n = 21) | 7 | 2 | 4
Delayed surgery followed by radiation therapy (n = 104) | 16 | 6 | 8
Delayed surgery alone (n = 48) | 8 | 3 | 8
No local treatment (n = 16) | 12 | 4 | 0
Preoperative radiation therapy followed by delayed surgery (n = 20) | 4 | 0 | 6

EpSSG = European paediatric Soft Tissue Sarcoma Study Group; No. = number; NRSTS = nonrhabdomyosarcomatous soft tissue sarcomas.

^a^Adapted from Ferrari et al.[87]

The authors concluded that adjuvant therapy (radiation therapy and chemotherapy) could safely be omitted in the group of patients assigned to surgery alone. Their criteria included the following:[87]

- Synovial cell: Intergroup Rhabdomyosarcoma Study (IRS) group I tumor size <5 cm.
- Adult-type NRSTS: IRS group I tumor size <5 cm, any grade.
- Adult-type NRSTS: IRS group I tumor size >5 cm, tumor grade I.
- Adult-type NRSTS: IRS group II any tumor size, tumor grade I.

They also concluded that improving the outcome for patients with high-risk, initially resected, adult-type NRSTS and those with initially unresected disease remains a major clinical challenge.[87]

In a pooled analysis from U.S. and European pediatric centers, outcomes were better for patients whose tumor removal procedure was deemed complete than for patients whose tumor removal was incomplete. Outcomes were better for patients who received radiation therapy than for patients who did not.[84][Level of evidence C1]

Because long-term morbidity must be minimized while disease-free survival is maximized, the ideal therapy for each patient must be carefully and individually determined using these prognostic factors before initiating therapy.[29,88-92]

### References

Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Hawkins DS, Black JO, Orbach D, et al.: Nonrhabdomyosarcoma soft-tissue sarcomas. In: Blaney SM, Helman LJ, Adamson PC, eds.: Pizzo and Poplack's Pediatric Oncology. 8th ed. Wolters Kluwer, 2020, pp 721-46.
Surveillance, Epidemiology, and End Results (SEER) Program: SEER*Stat Database: Incidence - SEER 18 Regs Research Data + Hurricane Katrina Impacted Louisiana Cases, Nov 2017 Sub (1973-2015 varying) - Linked To County Attributes - Total U.S., 1969-2016 Counties [Database]. National Cancer Institute, DCCPS, Surveillance Research Program, released April 2018, based on the November 2017 submission. Available online (https://seer.cancer.gov/data/). Last accessed October 12, 2022.
Weiss SW, Goldblum JR: General considerations. In: Weiss SW, Goldblum JR: Enzinger and Weiss's Soft Tissue Tumors. 5th ed. Mosby, 2008, pp 1-14.
Ferrari A, Sultan I, Huang TT, et al.: Soft tissue sarcoma across the age spectrum: a population-based study from the Surveillance Epidemiology and End Results database. Pediatr Blood Cancer 57 (6): 943-9, 2011.21793180
Chang F, Syrjänen S, Syrjänen K: Implications of the p53 tumor-suppressor gene in clinical oncology. J Clin Oncol 13 (4): 1009-22, 1995.7707100 95222299
Plon SE, Malkin D: Childhood cancer and hereditary. In: Pizzo PA, Poplack DG, eds.: Principles and Practice of Pediatric Oncology. 7th ed. Lippincott Williams and Wilkins, 2015, pp 13-31.
Groen EJ, Roos A, Muntinghe FL, et al.: Extra-intestinal manifestations of familial adenomatous polyposis. Ann Surg Oncol 15 (9): 2439-50, 2008.18612695
Kleinerman RA, Tucker MA, Abramson DH, et al.: Risk of soft tissue sarcomas by individual subtype in survivors of hereditary retinoblastoma. J Natl Cancer Inst 99 (1): 24-31, 2007.17202110
Wong JR, Morton LM, Tucker MA, et al.: Risk of subsequent malignant neoplasms in long-term hereditary retinoblastoma survivors after chemotherapy and radiotherapy. J Clin Oncol 32 (29): 3284-90, 2014.25185089
Eaton KW, Tooke LS, Wainwright LM, et al.: Spectrum of SMARCB1/INI1 mutations in familial and sporadic rhabdoid tumors. Pediatr Blood Cancer 56 (1): 7-15, 2011.21108436
Weiss SW, Goldblum JR: Benign tumors of peripheral nerves. In: Weiss SW, Goldblum JR: Enzinger and Weiss's Soft Tissue Tumors. 5th ed. Mosby, 2008, pp 825-901.
deCou JM, Rao BN, Parham DM, et al.: Malignant peripheral nerve sheath tumors: the St. Jude Children's Research Hospital experience. Ann Surg Oncol 2 (6): 524-9, 1995.8591083 96126398
Stark AM, Buhl R, Hugo HH, et al.: Malignant peripheral nerve sheath tumours--report of 8 cases and review of the literature. Acta Neurochir (Wien) 143 (4): 357-63; discussion 363-4, 2001.11437289 21330289
Goto M, Miller RW, Ishikawa Y, et al.: Excess of rare cancers in Werner syndrome (adult progeria). Cancer Epidemiol Biomarkers Prev 5 (4): 239-46, 1996.8722214
Fricke BL, Donnelly LF, Casper KA, et al.: Frequency and imaging appearance of hepatic angiomyolipomas in pediatric and adult patients with tuberous sclerosis. AJR Am J Roentgenol 182 (4): 1027-30, 2004.15039181
Adriaensen ME, Schaefer-Prokop CM, Duyndam DA, et al.: Radiological evidence of lymphangioleiomyomatosis in female and male patients with tuberous sclerosis complex. Clin Radiol 66 (7): 625-8, 2011.21459371
Hornick JL, Fletcher CD: PEComa: what do we know so far? Histopathology 48 (1): 75-82, 2006.16359539
Kesserwan C, Sokolic R, Cowen EW, et al.: Multicentric dermatofibrosarcoma protuberans in patients with adenosine deaminase-deficient severe combined immune deficiency. J Allergy Clin Immunol 129 (3): 762-769.e1, 2012.22153773
Spunt SL, Million L, Coffin C: The nonrhabdomyosarcoma soft tissue sarcoma. In: Pizzo PA, Poplack DG, eds.: Principles and Practice of Pediatric Oncology. 7th ed. Lippincott Williams and Wilkins, 2015, pp 827-54.
Weiss SW, Goldblum JR: Malignant fibrous histiocytoma (pleomorphic undifferentiated sarcoma). In: Weiss SW, Goldblum JR: Enzinger and Weiss's Soft Tissue Tumors. 5th ed. Mosby, 2008, pp 403-27.
Tukenova M, Guibout C, Hawkins M, et al.: Radiation therapy and late mortality from second sarcoma, carcinoma, and hematological malignancies after a solid cancer in childhood. Int J Radiat Oncol Biol Phys 80 (2): 339-46, 2011.20646844
Bartkowiak D, Humble N, Suhr P, et al.: Second cancer after radiotherapy, 1981-2007. Radiother Oncol 105 (1): 122-6, 2012.21993405
Casey DL, Friedman DN, Moskowitz CS, et al.: Second cancer risk in childhood cancer survivors treated with intensity-modulated radiation therapy (IMRT). Pediatr Blood Cancer 62 (2): 311-316, 2015.25328040
McClain KL, Leach CT, Jenson HB, et al.: Association of Epstein-Barr virus with leiomyosarcomas in children with AIDS. N Engl J Med 332 (1): 12-8, 1995.7990860 95082833
Dillon P, Maurer H, Jenkins J, et al.: A prospective study of nonrhabdomyosarcoma soft tissue sarcomas in the pediatric age group. J Pediatr Surg 27 (2): 241-4; discussion 244-5, 1992.1314309 92226934
Rao BN: Nonrhabdomyosarcoma in children: prognostic factors influencing survival. Semin Surg Oncol 9 (6): 524-31, 1993 Nov-Dec.8284572 94112439
Zeytoonjian T, Mankin HJ, Gebhardt MC, et al.: Distal lower extremity sarcomas: frequency of occurrence and patient survival rate. Foot Ankle Int 25 (5): 325-30, 2004.15134614
Benesch M, von Bueren AO, Dantonello T, et al.: Primary intracranial soft tissue sarcoma in children and adolescents: a cooperative analysis of the European CWS and HIT study groups. J Neurooncol 111 (3): 337-45, 2013.23229762
Weiss SW, Goldblum JR: Miscellaneous tumors of intermediate malignancy. In: Weiss SW, Goldblum JR: Enzinger and Weiss's Soft Tissue Tumors. 5th ed. Mosby, 2008, pp 1093-1160.
Giraudo C, Schoot R, Cardoen L, et al.: Indeterminate pulmonary nodules in non-rhabdomyosarcoma soft tissue sarcoma: A study of the European paediatric Soft Tissue Sarcoma Study Group. Cancer 130 (4): 597-608, 2024.37846799
Mody RJ, Bui C, Hutchinson RJ, et al.: FDG PET imaging of childhood sarcomas. Pediatr Blood Cancer 54 (2): 222-7, 2010.19890901
Tateishi U, Hosono A, Makimoto A, et al.: Accuracy of 18F fluorodeoxyglucose positron emission tomography/computed tomography in staging of pediatric sarcomas. J Pediatr Hematol Oncol 29 (9): 608-12, 2007.17805034
Sargar K, Kao SC, Spunt SL, et al.: MRI and CT of Low-Grade Fibromyxoid Sarcoma in Children: A Report From Children's Oncology Group Study ARST0332. AJR Am J Roentgenol 205 (2): 414-20, 2015.26204295
Weiss SW, Goldblum JR: Enzinger and Weiss's Soft Tissue Tumors. 5th ed. Mosby, 2008.
Recommendations for the reporting of soft tissue sarcomas. Association of Directors of Anatomic and Surgical Pathology. Mod Pathol 11 (12): 1257-61, 1998.9872660 99087695
Strauss DC, Qureshi YA, Hayes AJ, et al.: The role of core needle biopsy in the diagnosis of suspected soft tissue tumours. J Surg Oncol 102 (5): 523-9, 2010.20872955
Chowdhury T, Barnacle A, Haque S, et al.: Ultrasound-guided core needle biopsy for the diagnosis of rhabdomyosarcoma in childhood. Pediatr Blood Cancer 53 (3): 356-60, 2009.19418540
Tuttle R, Kane JM: Biopsy techniques for soft tissue and bowel sarcomas. J Surg Oncol 111 (5): 504-12, 2015.25663366
Coffin CM, Dehner LP, O'Shea PA: Pediatric Soft Tissue Tumors: A Clinical, Pathological, and Therapeutic Approach. Williams and Wilkins, 1997.
Smith LM, Watterson J, Scott SM: Medical and surgical management of pediatric soft tissue tumors. In: Coffin CM, Dehner LP, O'Shea PA: Pediatric Soft Tissue Tumors: A Clinical, Pathological, and Therapeutic Approach. Williams and Wilkins, 1997, pp 360-71.
Neville HL, Andrassy RJ, Lally KP, et al.: Lymphatic mapping with sentinel node biopsy in pediatric patients. J Pediatr Surg 35 (6): 961-4, 2000.10873044 20329445
Neville HL, Raney RB, Andrassy RJ, et al.: Multidisciplinary management of pediatric soft-tissue sarcoma. Oncology (Huntingt) 14 (10): 1471-81; discussion 1482-6, 1489-90, 2000.11098512 20549994
Kayton ML, Delgado R, Busam K, et al.: Experience with 31 sentinel lymph node biopsies for sarcomas and carcinomas in pediatric patients. Cancer 112 (9): 2052-9, 2008.18338809
Dall'Igna P, De Corti F, Alaggio R, et al.: Sentinel node biopsy in pediatric patients: the experience in a single institution. Eur J Pediatr Surg 24 (6): 482-7, 2014.25478665
Parida L, Morrisson GT, Shammas A, et al.: Role of lymphoscintigraphy and sentinel lymph node biopsy in the management of pediatric melanoma and sarcoma. Pediatr Surg Int 28 (6): 571-8, 2012.22526545
Alcorn KM, Deans KJ, Congeni A, et al.: Sentinel lymph node biopsy in pediatric soft tissue sarcoma patients: utility and concordance with imaging. J Pediatr Surg 48 (9): 1903-6, 2013.24074665
Wagner LM, Kremer N, Gelfand MJ, et al.: Detection of lymph node metastases in pediatric and adolescent/young adult sarcoma: Sentinel lymph node biopsy versus fludeoxyglucose positron emission tomography imaging-A prospective trial. Cancer 123 (1): 155-160, 2017.27563842
Alvarez E, He J, Spunt SL, et al.: Lymph node metastases in paediatric and young adult patients with non-rhabdomyosarcoma soft tissue sarcoma (NRSTS): Findings from Children's Oncology Group (COG) study ARST0332. Eur J Cancer 180: 89-98, 2023.36566574
Chui CH, Spunt SL, Liu T, et al.: Is reexcision in pediatric nonrhabdomyosarcoma soft tissue sarcoma necessary after an initial unplanned resection? J Pediatr Surg 37 (10): 1424-9, 2002.12378447
Cecchetto G, Guglielmi M, Inserra A, et al.: Primary re-excision: the Italian experience in patients with localized soft-tissue sarcomas. Pediatr Surg Int 17 (7): 532-4, 2001.11666052 21522149
Qureshi YA, Huddy JR, Miller JD, et al.: Unplanned excision of soft tissue sarcoma results in increased rates of local recurrence despite full further oncological treatment. Ann Surg Oncol 19 (3): 871-7, 2012.21792512
Sandberg AA: Translocations in malignant tumors. Am J Pathol 159 (6): 1979-80, 2001.11733346 21590018
Slater O, Shipley J: Clinical relevance of molecular genetics to paediatric sarcomas. J Clin Pathol 60 (11): 1187-94, 2007.17468291
Mertens F, Antonescu CR, Hohenberger P, et al.: Translocation-related sarcomas. Semin Oncol 36 (4): 312-23, 2009.19664492
Romeo S, Dei Tos AP: Clinical application of molecular pathology in sarcomas. Curr Opin Oncol 23 (4): 379-84, 2011.21577110
Schaefer IM, Cote GM, Hornick JL: Contemporary Sarcoma Diagnosis, Genetics, and Genomics. J Clin Oncol 36 (2): 101-110, 2018.29220288
Ladanyi M, Lui MY, Antonescu CR, et al.: The der(17)t(X;17)(p11;q25) of human alveolar soft part sarcoma fuses the TFE3 transcription factor gene to ASPL, a novel gene at 17q25. Oncogene 20 (1): 48-57, 2001.11244503 21140288
Ladanyi M: The emerging molecular genetics of sarcoma translocations. Diagn Mol Pathol 4 (3): 162-73, 1995.7493135 96043922
Williams A, Bartle G, Sumathi VP, et al.: Detection of ASPL/TFE3 fusion transcripts and the TFE3 antigen in formalin-fixed, paraffin-embedded tissue in a series of 18 cases of alveolar soft part sarcoma: useful diagnostic tools in cases with unusual histological features. Virchows Arch 458 (3): 291-300, 2011.21279521
Antonescu CR, Dal Cin P, Nafa K, et al.: EWSR1-CREB1 is the predominant gene fusion in angiomatoid fibrous histiocytoma. Genes Chromosomes Cancer 46 (12): 1051-60, 2007.17724745
Hisaoka M, Ishida T, Kuo TT, et al.: Clear cell sarcoma of soft tissue: a clinicopathologic, immunohistochemical, and molecular analysis of 33 cases. Am J Surg Pathol 32 (3): 452-60, 2008.18300804
Barnoud R, Sabourin JC, Pasquier D, et al.: Immunohistochemical expression of WT1 by desmoplastic small round cell tumor: a comparative study with other small round cell tumors. Am J Surg Pathol 24 (6): 830-6, 2000.10843285 20300271
Wang LL, Perlman EJ, Vujanic GM, et al.: Desmoplastic small round cell tumor of the kidney in childhood. Am J Surg Pathol 31 (4): 576-84, 2007.17414105
Errani C, Zhang L, Sung YS, et al.: A novel WWTR1-CAMTA1 gene fusion is a consistent abnormality in epithelioid hemangioendothelioma of different anatomic sites. Genes Chromosomes Cancer 50 (8): 644-53, 2011.21584898
Haller F, Knopf J, Ackermann A, et al.: Paediatric and adult soft tissue sarcomas with NTRK1 gene fusions: a subset of spindle cell sarcomas unified by a prominent myopericytic/haemangiopericytic pattern. J Pathol 238 (5): 700-10, 2016.26863915
Jain S, Xu R, Prieto VG, et al.: Molecular classification of soft tissue sarcomas and its clinical applications. Int J Clin Exp Pathol 3 (4): 416-28, 2010.20490332
Mariño-Enríquez A, Wang WL, Roy A, et al.: Epithelioid inflammatory myofibroblastic sarcoma: An aggressive intra-abdominal variant of inflammatory myofibroblastic tumor with nuclear membrane or perinuclear ALK. Am J Surg Pathol 35 (1): 135-44, 2011.21164297
Lovly CM, Gupta A, Lipson D, et al.: Inflammatory myofibroblastic tumors harbor multiple potentially actionable kinase fusions. Cancer Discov 4 (8): 889-95, 2014.24875859
Agaimy A, Bieg M, Michal M, et al.: Recurrent Somatic PDGFRB Mutations in Sporadic Infantile/Solitary Adult Myofibromas But Not in Angioleiomyomas and Myopericytomas. Am J Surg Pathol 41 (2): 195-203, 2017.27776010
Spunt SL, Hill DA, Motosue AM, et al.: Clinical features and outcome of initially unresected nonmetastatic pediatric nonrhabdomyosarcoma soft tissue sarcoma. J Clin Oncol 20 (15): 3225-35, 2002.12149295 22144286
Spunt SL, Poquette CA, Hurt YS, et al.: Prognostic factors for children and adolescents with surgically resected nonrhabdomyosarcoma soft tissue sarcoma: an analysis of 121 patients treated at St Jude Children's Research Hospital. J Clin Oncol 17 (12): 3697-705, 1999.10577841
Ferrari A, Casanova M, Collini P, et al.: Adult-type soft tissue sarcomas in pediatric-age patients: experience at the Istituto Nazionale Tumori in Milan. J Clin Oncol 23 (18): 4021-30, 2005.15767645
Brooks AD, Heslin MJ, Leung DH, et al.: Superficial extremity soft tissue sarcoma: an analysis of prognostic factors. Ann Surg Oncol 5 (1): 41-7, 1998 Jan-Feb.9524707 98185395
Ferrari A, Miceli R, Meazza C, et al.: Soft tissue sarcomas of childhood and adolescence: the prognostic role of tumor size in relation to patient body size. J Clin Oncol 27 (3): 371-6, 2009.19064986
Rodeberg DA, Stoner JA, Garcia-Henriquez N, et al.: Tumor volume and patient weight as predictors of outcome in children with intermediate risk rhabdomyosarcoma: a report from the Children's Oncology Group. Cancer 117 (11): 2541-50, 2011.24048802
Hong DS, DuBois SG, Kummar S, et al.: Larotrectinib in patients with TRK fusion-positive solid tumours: a pooled analysis of three phase 1/2 clinical trials. Lancet Oncol 21 (4): 531-540, 2020.32105622
Weiss SW, Goldblum JR: Enzinger and Weiss's Soft Tissue Tumors. 4th ed. Mosby, 2001.
Spunt SL, Million L, Chi YY, et al.: A risk-based treatment strategy for non-rhabdomyosarcoma soft-tissue sarcomas in patients younger than 30 years (ARST0332): a Children's Oncology Group prospective study. Lancet Oncol 21 (1): 145-161, 2020.31786124
Million L, Hayes-Jordan A, Chi YY, et al.: Local Control For High-Grade Nonrhabdomyosarcoma Soft Tissue Sarcoma Assigned to Radiation Therapy on ARST0332: A Report From the Childrens Oncology Group. Int J Radiat Oncol Biol Phys 110 (3): 821-830, 2021.33548339
O'Sullivan B, Davis AM, Turcotte R, et al.: Preoperative versus postoperative radiotherapy in soft-tissue sarcoma of the limbs: a randomised trial. Lancet 359 (9325): 2235-41, 2002.12103287 22100115
Ferrari A, Miceli R, Rey A, et al.: Non-metastatic unresected paediatric non-rhabdomyosarcoma soft tissue sarcomas: results of a pooled analysis from United States and European groups. Eur J Cancer 47 (5): 724-31, 2011.21145727
Smith KB, Indelicato DJ, Knapik JA, et al.: Definitive radiotherapy for unresectable pediatric and young adult nonrhabdomyosarcoma soft tissue sarcoma. Pediatr Blood Cancer 57 (2): 247-51, 2011.21671361
Ferrari A, Magni C, Bergamaschi L, et al.: Pediatric nonrhabdomyosarcoma soft tissue sarcomas arising at visceral sites. Pediatr Blood Cancer 64 (9): , 2017.28233470
Ferrari A, van Noesel MM, Brennan B, et al.: Paediatric non-rhabdomyosarcoma soft tissue sarcomas: the prospective NRSTS 2005 study by the European Pediatric Soft Tissue Sarcoma Study Group (EpSSG). Lancet Child Adolesc Health 5 (8): 546-558, 2021.34214481
Dillon PW, Whalen TV, Azizkhan RG, et al.: Neonatal soft tissue sarcomas: the influence of pathology on treatment and survival. Children's Cancer Group Surgical Committee. J Pediatr Surg 30 (7): 1038-41, 1995.7472928 96070553
Pappo AS, Fontanesi J, Luo X, et al.: Synovial sarcoma in children and adolescents: the St Jude Children's Research Hospital experience. J Clin Oncol 12 (11): 2360-6, 1994.7964951 95054260
Marcus KC, Grier HE, Shamberger RC, et al.: Childhood soft tissue sarcoma: a 20-year experience. J Pediatr 131 (4): 603-7, 1997.9386667 98047898
Pratt CB, Pappo AS, Gieser P, et al.: Role of adjuvant chemotherapy in the treatment of surgically resected pediatric nonrhabdomyosarcomatous soft tissue sarcomas: A Pediatric Oncology Group Study. J Clin Oncol 17 (4): 1219, 1999.10561182 20029911
Pratt CB, Maurer HM, Gieser P, et al.: Treatment of unresectable or metastatic pediatric soft tissue sarcomas with surgery, irradiation, and chemotherapy: a Pediatric Oncology Group study. Med Pediatr Oncol 30 (4): 201-9, 1998.9473754 98134023

## Histopathological Classification of Childhood Soft Tissue Sarcoma

### World Health Organization (WHO) Classification of Soft Tissue Tumors

The WHO classification system for cancer represents the common nomenclature for cancer worldwide. In the United States, it has been adopted by the American Joint Committee on Cancer (AJCC) for sarcoma staging and the College of American Pathologists (CAP) cancer protocols for bone and soft tissue sarcomas. The WHO published a revision to their classification of soft tissue and bone tumors in 2020. The classification had several updates to existing classification, nomenclature, grading, and risk stratification schemes. The revised classification includes newly described entities, and it uses molecular alterations in the classifications.[1]

The grading of soft tissue tumors has always been a controversial issue. The 2020 WHO classification represents the consensus of several soft tissue pathologists and geneticists, as well as a medical oncologist, radiologist, and surgeon. This edition further integrates morphological and genetic information into the classification. For example, a new category of tumors called NTRK-rearranged spindle cell neoplasms was included, but infantile fibrosarcoma was excluded from this group. Ewing sarcoma was removed from the bone tumor section and, instead, is in the undifferentiated small cell sarcomas of bone and soft tissue section. This classification reflects the variable presentation sites and the variety of translocations seen in Ewing sarcoma. This classification also separated Ewing sarcoma from entities such as CIC-rearranged sarcomas, BCOR-rearranged sarcomas, and EWSR1 gene fusions involving non-ETS partner genes.[1]

1. Adipocytic tumors.
  a. Benign.
    - Lipoma not otherwise specified (NOS).
    - Lipomatosis.
    - Lipomatosis of nerve.
    - Lipoblastomatosis.
    - Angiolipoma NOS.
    - Myolipoma.
    - Chondroid lipoma.
    - Spindle cell lipoma.
    - Atypical spindle cell/pleomorphic lipomatous tumor.
    - Hibernoma.
  b. Intermediate (locally aggressive).
    - Atypical lipomatous tumor.
  c. Malignant.
    - Liposarcoma, well-differentiated, NOS.
    - Dedifferentiated liposarcoma.
    - Myxoid liposarcoma.
    - Pleomorphic liposarcoma.
    - Myxoid pleomorphic liposarcoma.
2. Chondro-osseous tumors.
  a. Benign.
    - Chondroma NOS.
  b. Malignant.
    - Osteosarcoma, extraskeletal.
3. Fibroblastic and myofibroblastic tumors.
  a. Benign.
    - Nodular fasciitis.
    - Proliferative fasciitis.
    - Proliferative myositis.
    - Myositis ossificans and fibro-osseous pseudotumor of digits.
    - Ischemic fasciitis.
    - Elastofibroma.
    - Fibrous hamartoma of infancy.
    - Fibromatosis colli.
    - Juvenile hyaline fibromatosis.
    - Inclusion body fibromatosis.
    - Fibroma of tendon sheath.
    - Desmoplastic fibroblastoma.
    - Myofibroblastoma.
    - Calcifying aponeurotic fibroma.
    - EWSR1::SMAD3-positive fibroblastic tumor (emerging).
    - Angiomyofibroblastoma.
    - Cellular angiofibroma.
    - Angiofibroma NOS.
    - Nuchal fibroma.
    - Acral fibromyxoma.
    - Gardner fibroma.
  b. Intermediate (locally aggressive).
    - Solitary fibrous tumor, benign.
    - Palmar/plantar-type fibromatosis.
    - Desmoid-type fibromatosis (previously called desmoid tumor or aggressive fibromatoses).
    - Lipofibromatosis.
    - Giant cell fibroblastoma.
  c. Intermediate (rarely metastasizing).
    - Dermatofibrosarcoma protuberans NOS.
      - Pigmented dermatofibrosarcoma protuberans.
      - Dermatofibrosarcoma protuberans, fibrosarcomatous.
      - Myxoid dermatofibrosarcoma protuberans.
      - Plaque-like dermatofibrosarcoma protuberans.
    - Solitary fibrous tumor NOS.
    - Inflammatory myofibroblastic tumor.
      - Epithelioid inflammatory myofibroblastic sarcoma.
    - Myofibroblastic sarcoma.
    - Superficial CD34-positive fibroblastic tumor.
    - Myxoinflammatory fibroblastic sarcoma.
    - Infantile fibrosarcoma.[2]
  d. Malignant.
    - Solitary fibrous tumor, malignant.
    - Fibrosarcoma NOS.
    - Myxofibrosarcoma.
    - Low-grade fibromyxoid sarcoma.[3]
    - Sclerosing epithelioid fibrosarcoma.
4. Skeletal muscle tumors.
  a. Benign.
    - Rhabdomyoma NOS.
  b. Malignant.
    - Rhabdomyosarcoma (embryonal, spindle cell/sclerosing, alveolar, and pleomorphic forms). For more information, see Childhood Rhabdomyosarcoma Treatment.
    - Ectomesenchymoma.
5. Smooth muscle tumors.
  a. Benign and intermediate.
    - Leiomyoma NOS.
    - Smooth muscle tumor of uncertain malignant potential.
  b. Malignant.
    - Leiomyosarcoma NOS.
    Angioleiomyoma was reclassified under perivascular tumors.
6. So-called fibrohistiocytic tumors.
  a. Benign.
    - Tenosynovial giant cell tumor NOS.
      - Diffuse type.
    - Deep benign fibrous histiocytoma.
  b. Intermediate (rarely metastasizing).
    - Plexiform fibrohistiocytic tumor.
    - Giant cell tumor of soft parts NOS.
  c. Malignant.
    - Malignant tenosynovial giant cell tumor.
7. Peripheral nerve sheath tumors.
  a. Benign.
    - Schwannoma NOS (including variants).
    - Neurofibroma NOS (including variants).
      - Plexiform neurofibroma.
    - Perineurioma NOS.
    - Granular cell tumor NOS.
    - Nerve sheath myxoma.
    - Solitary circumscribed neuroma.
    - Meningioma NOS.
    - Benign triton tumor/neuromuscular choristoma.
    - Hybrid nerve sheath tumor.
  b. Malignant.
    - Malignant peripheral nerve sheath tumor NOS.
      - Malignant peripheral nerve sheath tumor, epithelioid.
    - Melanotic malignant peripheral nerve sheath tumor.
    - Granular cell tumor, malignant.
    - Perineurioma, malignant.
8. Pericytic (perivascular) tumors.
  a. Benign and intermediate.
    - Glomus tumor NOS (including variants).
      - Glomangiomatosis.
    - Myopericytoma.
      - Myofibromatosis.
      - Myofibroma (hemangiopericytomas are now included in recent WHO classification).
      - Infantile myofibromatosis.
    - Angioleiomyoma.
  b. Malignant.
    - Glomus tumor, malignant.
9. Tumors of uncertain differentiation.
  a. Benign.
    - Myxoma NOS.
    - Aggressive angiomyxoma.
    - Pleomorphic hyalinizing angiectatic tumor.
    - Phosphaturic mesenchymal tumor NOS.
    - Perivascular epithelioid tumor, benign.
    - Angiomyolipoma.
  b. Intermediate (locally aggressive).
    - Hemosiderotic fibrolipomatous tumor.
    - Angiomyolipoma, epithelioid.
  c. Intermediate (rarely metastasizing).
    - Atypical fibroxanthoma.
    - Angiomatoid fibrous histiocytoma.
    - Ossifying fibromyxoid tumor NOS.
    - Mixed tumor NOS.
    - Mixed tumor, malignant, NOS.
    - Myoepithelioma NOS.
  d. Malignant.
    - Phosphaturic mesenchymal tumor, malignant.
    - NTRK-rearranged spindle cell neoplasm (emerging).
    - Synovial sarcoma NOS.
      - Synovial sarcoma, spindle cell.
      - Synovial sarcoma, biphasic.
      - Synovial sarcoma, poorly differentiated.
    - Epithelioid sarcoma.
    - Alveolar soft part sarcoma.
    - Clear cell sarcoma NOS.
    - Extraskeletal myxoid chondrosarcoma.
    - Desmoplastic small round cell tumor.
    - Rhabdoid tumor NOS (extrarenal).
    - Perivascular epithelioid tumor, malignant.
    - Intimal sarcoma.
    - Ossifying fibromyxoid tumor, malignant.
    - Myoepithelial carcinoma.
    - Undifferentiated sarcoma.
    - Spindle cell sarcoma, undifferentiated.
    - Pleomorphic sarcoma, undifferentiated.
    - Intracranial mesenchymal tumor.
    - Round cell sarcoma, undifferentiated.
10. Vascular tumors.
  a. Benign.
    - Hemangioma NOS. For more information, see Childhood Vascular Tumors Treatment.
    - Intramuscular hemangioma.
    - Arteriovenous hemangioma.
    - Venous hemangioma.
    - Epithelioid hemangioma.
    - Lymphangioma NOS.
    - Cystic lymphangioma.
    - Acquired tufted hemangioma.
  b. Intermediate (locally aggressive).
    - Kaposiform hemangioendothelioma.
  c. Intermediate (rarely metastasizing).
    - Retiform hemangioendothelioma.
    - Papillary intralymphatic angioendothelioma.
    - Composite hemangioendothelioma.
    - Kaposi sarcoma.
      - Classic indolent Kaposi sarcoma.
      - Endemic African Kaposi sarcoma.
      - AIDS-associated Kaposi sarcoma.
      - Iatrogenic Kaposi sarcoma.
    - Pseudomyogenic (epithelioid sarcoma-like) hemangioendothelioma.
  d. Malignant.
    - Epithelioid hemangioendothelioma NOS.
      - Epithelioid hemangioendothelioma with WWTR1::CAMTA1 fusion.
      - Epithelioid hemangioendothelioma with YAP1::TFE3 fusion.
    - Angiosarcoma.

With the increased use of next-generation sequencing techniques and heightened awareness of recently approved tyrosine kinase inhibitors that target NTRK and other genes, newer subgroups of pediatric soft tissue lesions that are characterized by kinase fusions have been identified and share a similar morphological spectrum. Identifying these rare entities is important because some of them might be amenable to therapeutic targeting with novel agents. Some examples of these lesions are described below.[4]

- Lipofibromatosis-like neural tumors are superficial tumors that commonly affect children, and the cells are immunoreactive for S100. These tumors commonly have NTRK1 fusions but rarely harbor RET or ALK fusions.
- Spindle cell tumors with S100 and CD34 positivity that resemble intermediate-grade malignant peripheral nerve sheath tumors predominate in children and young adults and can affect bone and soft tissues. They have fusions in various genes, including RAF1, BRAF, NTRK1, and NTRK2.
- Infantile fibrosarcoma–like lesions morphologically resemble infantile fibrosarcoma and most commonly affect patients younger than 2 years. They have a predilection for intraabdominal sites. They often exhibit alternate fusions, involving genes such as BRAF, NTRK1, and MET.
- Spindle cell sarcomas with hemangiopericytic and myopericytic patterns can affect children and have NTRK1 fusions.
- RAF1 fusion–positive spindle cell sarcomas can be seen in children and adults and often arise in the trunk. They rarely behave aggressively.
- BRAF fusion–positive soft tissue tumors have been associated with infantile fibrosarcoma–like variants or spindle cell sarcomas that resemble malignant peripheral nerve sheath tumors. They have been reported in children and often involve the abdominal cavity.
- RET fusion–positive tumors predominantly affect children and have a similar phenotype to NTRK fusion–positive tumors. They can display fibroblastic and neural-like differentiation. These tumors are sensitive to the highly selective small-molecule RET inhibitor selpercatinib.[5]

### References

WHO Classification of Tumours Editorial Board: WHO Classification of Tumours. Volume 3: Soft Tissue and Bone Tumours. 5th ed., IARC Press, 2020.
Steelman C, Katzenstein H, Parham D, et al.: Unusual presentation of congenital infantile fibrosarcoma in seven infants with molecular-genetic analysis. Fetal Pediatr Pathol 30 (5): 329-37, 2011.21843073
Evans HL: Low-grade fibromyxoid sarcoma: a clinicopathologic study of 33 cases with long-term follow-up. Am J Surg Pathol 35 (10): 1450-62, 2011.21921785
Antonescu CR: Emerging soft tissue tumors with kinase fusions: An overview of the recent literature with an emphasis on diagnostic criteria. Genes Chromosomes Cancer 59 (8): 437-444, 2020.32243019
Ortiz MV, Gerdemann U, Raju SG, et al.: Activity of the Highly Specific RET Inhibitor Selpercatinib (LOXO-292) in Pediatric Patients With Tumors Harboring RET Gene Alterations. JCO Precis Oncol 4: , 2020.32923911

## Staging and Grading Systems for Childhood Soft Tissue Sarcoma

Assessment of disease extent has an important role in predicting the clinical outcome and determining the most effective therapy for pediatric soft tissue sarcomas. As yet, there is no well-accepted assessment system that is applicable to all childhood sarcomas. The system from the American Joint Committee on Cancer (AJCC) that is used for adults has not been validated in pediatric studies.

No standardized staging system for pediatric nonrhabdomyosarcomatous soft tissue sarcomas (NRSTS) exists, but two systems are currently used to assess disease extent:[1]

- Surgico-pathological group system: The surgico-pathological group system used by the Intergroup Rhabdomyosarcoma Study is based on the amount, or extent, of tumor that remains after initial surgery and whether the disease has metastasized. This group system was used in early pediatric trials.[2] For more information, see the Intergroup Rhabdomyosarcoma Study Clinical Group System section.
- TNM staging system: The TNM staging system is a collaborative effort between the AJCC (United States) and the International Union Against Cancer (worldwide). Staging is based on the extent of the tumor (T), the extent of spread to the lymph nodes (N), the presence of metastasis (M), and the tumor grade. For the staging of soft tissue sarcoma from the eighth edition of the AJCC Cancer Staging Manual, see Tables 6, 7, 8, and 9.[3-7] The last Children's Oncology Group (COG) trial used the sixth edition AJCC Cancer Staging Manual for soft tissue sarcoma (with central pathology review).[1] A review of children with NRSTS was performed with data from the Surveillance, Epidemiology, and End Results (SEER) Program and identified 941 patients between 1988 and 2007.[8] The COG risk stratification was validated in this cohort.

### Intergroup Rhabdomyosarcoma Study Clinical Group System

#### Nonmetastatic disease

- Group I: Localized tumor completely resected with histologically negative margins.
- Group II: Grossly resected tumor with microscopic residual tumor at the margin(s) and/or extension into regional lymph nodes.
  - Group IIA: Localized, grossly resected tumor with microscopic residual disease.
  - Group IIB: Regional disease with involved nodes completely resected with no microscopic disease. The most proximal (to the patient, most distal to the tumor) regional lymph node must be negative.
  - Group IIC: Regional disease with involved nodes grossly resected but with evidence of residual microscopic disease at the primary site and/or histologic involvement of the most proximal regional lymph node in the dissection.
- Group III: Localized tumor, incompletely resected, or biopsy only, with gross residual tumor.

#### Metastatic disease

- Group IV: Any localized or regional tumor with distant metastases present at the time of diagnosis. This includes the presence of malignant cells in effusions (pleural, peritoneal) and/or cerebrospinal fluid (rare).

#### Recurrent/progressive disease

- Any soft tissue sarcoma that recurs after initial treatment or progresses after radiation therapy, chemotherapy, or initial surgery.

### TNM Staging System

The eighth edition of the AJCC Cancer Staging Manual has designated staging by the four criteria of tumor size, nodal status, histological grade, and metastasis and by anatomical primary tumor site (head and neck; trunk and extremities; abdomen and thoracic visceral organs; retroperitoneum; and unusual histologies and sites) (see Tables 6, 7, 8, and 9).[3-7] For information about unusual histologies and sites, see the AJCC Cancer Staging Manual.[7]

Table 6. Definition of Primary Tumor (T) for Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum; Head and Neck; and Abdomen and Thoracic Visceral Organs^a^

T Category | Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum | Soft Tissue Sarcoma of the Head and Neck | Soft Tissue Sarcoma of the Abdomen and Thoracic Visceral Organs
TX | Primary tumor cannot be assessed. | Primary tumor cannot be assessed. | Primary tumor cannot be assessed.
T0 | No evidence of primary tumor.
T1 | Tumor ≤5 cm in greatest dimension. | Tumor ≤2 cm. | Organ confined.
T2 | Tumor >5 cm and ≤10 cm in greatest dimension. | Tumor >2 to ≤4 cm. | Tumor extension into tissue beyond organ.
T2a | | | Invades serosa or visceral peritoneum.
T2b | | | Extension beyond serosa (mesentery).
T3 | Tumor >10 cm and ≤15 cm in greatest dimension. | Tumor >4 cm. | Invades another organ.
T4 | Tumor >15 cm in greatest dimension. | Tumor with invasion of adjoining structures. | Multifocal involvement.
T4a | | Tumor with orbital invasion, skull base/dural invasion, invasion of central compartment viscera, involvement of facial skeleton, or invasion of pterygoid muscles. | Multifocal (2 sites).
T4b | | Tumor with brain parenchymal invasion, carotid artery encasement, prevertebral muscle invasion, or central nervous system involvement via perineural spread. | Multifocal (3–5 sites).
T4c | | | Multifocal (>5 sites).

^a^Adapted from O'Sullivan et al.,[3] Yoon et al.,[4] Raut et al.,[5] and Pollock et al.[6]

Table 7. Definition of Regional Lymph Node (N) for Soft Tissue Sarcoma of the Head and Neck; Trunk and Extremities; Abdomen and Thoracic Visceral Organs; and Retroperitoneum^a^

N0 | No regional lymph node metastasis or unknown lymph node status.^b^
N1 | Regional lymph node metastasis.^b^

^a^Adapted from O'Sullivan et al.,[3] Yoon et al.,[4] Raut et al.,[5] and Pollock et al.[6]

^b^For soft tissue sarcoma of the abdomen and thoracic visceral organs, N0 = no lymph node involvement or unknown lymph node status and N1 = lymph node involvement present.

Table 8. Definition of Distant Metastasis (M) for Soft Tissue Sarcoma of the Head and Neck; Trunk and Extremities; Abdomen and Thoracic Visceral Organs; and Retroperitoneum^a^

M0 | No distant metastasis.^b^
M1 | Distant metastasis.^b^

^a^Adapted from O'Sullivan et al.,[3] Yoon et al.,[4] Raut et al.,[5] and Pollock et al.[6]

^b^For soft tissue sarcoma of the abdomen and thoracic visceral organs, M0 = no metastases and M1 = metastases present.

Table 9. AJCC Prognostic Stage Groups for Soft Tissue Sarcoma of the Trunk, Extremities, and Retroperitoneum^a^

Stage | T | N | M | Grade
IA | T1 | N0 | M0 | G1, GX
IB | T2, T3, T4 | N0 | M0 | G1, GX
II | T1 | N0 | M0 | G2, G3
IIIA | T2 | N0 | M0 | G2, G3
IIIB | T3, T4 | N0 | M0 | G2, G3
IIIB/IV^b^ | Any T | N1 | M0 | Any G
IV | Any T | Any N | M1 | Any G

T = primary tumor; N = regional lymph node; M = distant metastasis.

^a^Adapted from Yoon et al. [4] and Pollock et al.[6]

^b^Stage IIIB for soft tissue sarcoma of the retroperitoneum; stage IV for soft tissue sarcoma of the trunk and extremities.

### Soft Tissue Sarcoma Tumor Pathological Grading System

In most cases of soft tissue sarcomas, accurate histopathological classification alone does not yield optimal information about their clinical behavior. Therefore, several histological parameters are evaluated in the grading process, including the following:

- Degree of cellularity.
- Cellular pleomorphism.
- Mitotic activity.
- Degree of necrosis.
- Invasive growth.

This process is used to improve the correlation between histological findings and clinical outcome.[9] In children, grading of soft tissue sarcoma is complicated by certain factors, such as prognosis, patient age, extent of surgical resection, and ability to metastasize. For example, children younger than 4 years with infantile fibrosarcoma and hemangiopericytoma have a good prognosis, and angiomatoid fibrous histiocytoma and dermatofibrosarcoma protuberans can recur locally if incompletely excised but usually do not metastasize.

Testing the validity of a grading system within the pediatric population is difficult because of the rarity of these neoplasms. In 1986, the Pediatric Oncology Group (POG) conducted a prospective study on pediatric NRSTS and devised the POG grading system. Analysis of outcomes for patients with localized NRSTS demonstrated that patients with grade 3 tumors fared significantly worse than those with grade 1 or grade 2 lesions. This finding suggests that this system can accurately predict the clinical behavior of NRSTS.[9-11]

The POG and Fédération Nationale des Centres de Lutte Contre Le Cancer (FNCLCC) grading systems have proven to be of prognostic value in pediatric and adult NRSTS.[12-16] The COG uses the FNCLCC clinically. In a study of 130 tumors from children and adolescents with NRSTS enrolled in three prospective clinical trials, a correlation was found between the POG-assigned grade and the FNCLCC-assigned grade. However, grading did not correlate in all cases; 44 patients whose tumors received discrepant grades (POG grade 3, FNCLCC grade 1 or 2) had outcomes between concurrent grade 3 and grades 1 and 2. A mitotic index of 10 or greater emerged as an important prognostic factor.[17]

The COG ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) trial compared the POG and FNCLCC pathological grading systems as part of a prospective risk-based strategy. The study found that, in addition to tumor depth and invasiveness, the FNCLCC grade was strongly associated with event-free survival and overall survival.[18] The closed COG ARST1321 (NCT02180867) (https://www.cancer.gov/clinicaltrials/NCT02180867) trial used the FNCLCC system to assign histological grade.

The FNCLCC Sarcoma Group is described below. The POG grading system is no longer used.

#### FNCLCC grading system

The FNCLCC histological grading system was developed for adults with soft tissue sarcoma. The purpose of the grading system is to predict which patients will develop metastasis and subsequently benefit from postoperative chemotherapy.[19,20] For information about the FNCLCC histological grading system for adults, see the FNCLCC histological grade section in Soft Tissue Sarcoma Treatment.

### References

American Joint Committee on Cancer: AJCC Cancer Staging Manual. 6th ed. Springer, 2002.
Maurer HM, Beltangady M, Gehan EA, et al.: The Intergroup Rhabdomyosarcoma Study-I. A final report. Cancer 61 (2): 209-20, 1988.3275486 88079880
O'Sullivan B, Maki RG, Agulnik M, et al.: Soft tissue sarcoma of the head and neck. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 499-505.
Yoon SS, Maki RG, Asare EA, et al.: Soft tissue sarcoma of the trunk and extremities. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 507-15.
Raut CP, Maki RG, Baldini EH, et al.: Soft tissue sarcoma of the abdomen and thoracic visceral organs. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 517-21.
Pollock RE, Maki RG, Baldini EH, et al.: Soft tissue sarcoma of the retroperitoneum. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 531-7.
Maki RG, Folpe AL, Guadagnolo BA, et al.: Soft tissue sarcoma - unusual histologies and sites. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 539-45.
Waxweiler TV, Rusthoven CG, Proper MS, et al.: Non-Rhabdomyosarcoma Soft Tissue Sarcomas in Children: A Surveillance, Epidemiology, and End Results Analysis Validating COG Risk Stratifications. Int J Radiat Oncol Biol Phys 92 (2): 339-48, 2015.25968827
Parham DM, Webber BL, Jenkins JJ, et al.: Nonrhabdomyosarcomatous soft tissue sarcomas of childhood: formulation of a simplified system for grading. Mod Pathol 8 (7): 705-10, 1995.8539226 96077798
Recommendations for the reporting of soft tissue sarcomas. Association of Directors of Anatomic and Surgical Pathology. Mod Pathol 11 (12): 1257-61, 1998.9872660 99087695
Skytting B, Meis-Kindblom JM, Larsson O, et al.: Synovial sarcoma--identification of favorable and unfavorable histologic types: a Scandinavian sarcoma group study of 104 cases. Acta Orthop Scand 70 (6): 543-54, 1999.10665717 20127483
Rao BN: Nonrhabdomyosarcoma in children: prognostic factors influencing survival. Semin Surg Oncol 9 (6): 524-31, 1993 Nov-Dec.8284572 94112439
Pisters PW, Leung DH, Woodruff J, et al.: Analysis of prognostic factors in 1,041 patients with localized soft tissue sarcomas of the extremities. J Clin Oncol 14 (5): 1679-89, 1996.8622088 96208849
Coindre JM, Terrier P, Bui NB, et al.: Prognostic factors in adult patients with locally controlled soft tissue sarcoma. A study of 546 patients from the French Federation of Cancer Centers Sarcoma Group. J Clin Oncol 14 (3): 869-77, 1996.8622035 96186213
Pappo AS, Fontanesi J, Luo X, et al.: Synovial sarcoma in children and adolescents: the St Jude Children's Research Hospital experience. J Clin Oncol 12 (11): 2360-6, 1994.7964951 95054260
Pratt CB, Maurer HM, Gieser P, et al.: Treatment of unresectable or metastatic pediatric soft tissue sarcomas with surgery, irradiation, and chemotherapy: a Pediatric Oncology Group study. Med Pediatr Oncol 30 (4): 201-9, 1998.9473754 98134023
Khoury JD, Coffin CM, Spunt SL, et al.: Grading of nonrhabdomyosarcoma soft tissue sarcoma in children and adolescents: a comparison of parameters used for the Fédération Nationale des Centers de Lutte Contre le Cancer and Pediatric Oncology Group Systems. Cancer 116 (9): 2266-74, 2010.20166208
Spunt SL, Million L, Chi YY, et al.: A risk-based treatment strategy for non-rhabdomyosarcoma soft-tissue sarcomas in patients younger than 30 years (ARST0332): a Children's Oncology Group prospective study. Lancet Oncol 21 (1): 145-161, 2020.31786124
Coindre JM, Terrier P, Guillou L, et al.: Predictive value of grade for metastasis development in the main histologic types of adult soft tissue sarcomas: a study of 1240 patients from the French Federation of Cancer Centers Sarcoma Group. Cancer 91 (10): 1914-26, 2001.11346874 21244394
Guillou L, Coindre JM, Bonichon F, et al.: Comparative study of the National Cancer Institute and French Federation of Cancer Centers Sarcoma Group grading systems in a population of 410 adult patients with soft tissue sarcoma. J Clin Oncol 15 (1): 350-62, 1997.8996162

## Treatment Option Overview for Childhood Soft Tissue Sarcoma

Because of the rarity of pediatric nonrhabdomyosarcomatous soft tissue sarcomas (NRSTS), treatment should be coordinated by a multidisciplinary team that includes oncologists (pediatric or medical), pathologists, surgeons, and radiation oncologists for all children, adolescents, and young adults with these tumors. In addition, to better define the tumors' natural history and response to therapy, entry into national or institutional treatment protocols should be considered for children with rare neoplasms. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

The Children's Oncology Group (COG) performed a prospective nonrandomized trial (ARST0332 [NCT00346164] (https://www.cancer.gov/clinicaltrials/NCT00346164)) for patients with soft tissue sarcomas.[1]

Surgical resection of the primary tumor was classified as follows:

- R0 if the resection was complete with negative microscopic margins.
- R1 if the margins were microscopically positive.
- R2 if the resection left macroscopic residual tumor.

Patients were assigned to one of the following three risk groups:

1. Low risk: Nonmetastatic R0 or R1 low-grade, or ≤5 cm R1 high-grade tumor.
2. Intermediate risk: Nonmetastatic R0 or R1 >5 cm high-grade, or unresected tumor of any size or grade.
3. High risk: Metastatic tumor.

The treatment groups were as follows:

1. Surgery alone.
2. Radiation therapy (55.8 Gy).
3. Chemoradiation therapy (chemotherapy and 55.8 Gy radiation therapy).
4. Neoadjuvant chemoradiation therapy (chemotherapy and 45 Gy radiation therapy, then surgery and radiation therapy boost based on margins with continued chemotherapy).

Chemotherapy included six cycles of intravenous (IV) ifosfamide (3 g/m^2^ per dose) on days 1 through 3 and five cycles of IV doxorubicin (37.5 mg/m^2^ per dose) on days 1 to 2 every 3 weeks, with the sequence adjusted based on timing of surgery or radiation therapy.

The analysis included 529 evaluable patients: low risk (n = 222), intermediate risk (n = 227), and high risk (n = 80). Patients underwent surgery alone (n = 205), radiation therapy (n = 17), chemoradiation therapy (n = 111), and neoadjuvant chemoradiation therapy (n = 196).

At a median follow-up of 6.5 years (interquartile range [IQR], 4.9–7.9), the 5-year event-free survival (EFS) and overall survival (OS) rates, by risk group, were as follows:

- Low-risk group: EFS rate, 88.9% (95% confidence interval [CI], 84.0%–93.8%) and OS rate, 96.2% (95% CI, 93.2%–99.2%).
- Intermediate-risk group: EFS rate, 65.0% (95% CI, 58.2%–71.8%) and OS rate, 79.2% (95% CI, 73.4%–85.0%).
- High-risk group: EFS rate, 21.2% (95% CI, 11.4%–31.1%) and OS rate, 35.5% (95% CI, 23.6%–47.4%).

The authors concluded that pretreatment clinical features can be used to effectively define treatment failure risk and stratify young patients with NRSTS for risk-adapted therapy. Most low-risk patients can be cured without adjuvant therapy, avoiding known long-term treatment complications. Survival remains suboptimal for intermediate-risk and high-risk patients, and novel therapies are needed for these patients.

### Surgery

Surgical resection of the primary tumor is the predominant therapy for most NRSTS. In the COG ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) study, approximately 37% of patients younger than 30 years were treated with surgery alone.[1] Another 36% of patients had surgical resection after neoadjuvant chemoradiation therapy. Involvement of a surgeon with special expertise in the resection of soft tissue sarcomas is highly desirable.

After an appropriate biopsy and pathological diagnosis, every attempt is made to resect the primary tumor. Completeness of resection predicts outcome. In the COG ARST0332 study, complete resections with negative microscopic margins (R0) resulted in the best outcomes.[1]

- The 5-year EFS rates for patients treated with surgery and other modalities were the following:
  - 84% for patients who had R0 resections.
  - 66% for patients who had R1 resections.
  - 49% for patients who had R2 resections.
- The 5-year OS rates for patients treated with surgery and other modalities were the following:
  - 93% for patients who had R0 resections.
  - 80% for patients who had R1 resections.
  - 63% for patients who had R2 resections.
- The 5-year EFS rates for patients treated with surgery only were the following:
  - 96% for patients with low-grade tumors who had R0 resections.
  - 81% for patients with low-grade tumors who had R1 resections.
  - 84% for patients with high-grade tumors that were smaller than 5 cm and had R0 resections.

The COG reported results for the subset of patients with low-grade NRSTS enrolled in the ARST0332 study.[2] Low-risk patients were treated with surgery alone. Intermediate- and high-risk patients received ifosfamide/doxorubicin and radiation therapy, with definitive resection either before or after 12 weeks of chemotherapy and radiation therapy.

Table 10. Survival Results From the ARST0332 Study

Risk Group | 5-Year Event-Free Survival Rate | 5-Year Overall Survival Rate
Low risk | 90% | 100%
Intermediate risk | 55% | 78%
High risk | 25% | 25%

- In low-risk patients, local-only recurrences were seen in 10% of patients. No patients with margins of resection greater than 1 mm had local recurrences.
- Sixteen of 17 intermediate- and high-risk patients who completed neoadjuvant chemotherapy and radiation therapy underwent gross-total tumor resection, and 80% had negative margins.
- In the intermediate- and high-risk groups, events included one local recurrence and seven metastatic recurrences.

The timing of surgery depends on an assessment of the feasibility and morbidity of surgery. In the COG ARST0332 study, if the central review surgeon deemed the tumor unresectable without loss of limb, form, or function, the patient was treated in arm C with neoadjuvant radiation therapy. Surgery was performed 4 to 6 weeks after the completion of radiation therapy. This early surgery allowed for decreased morbidity, better wound healing, and more complete surgical resection. The outcomes in the COG ARST0332 study were nearly identical for intermediate-risk patients who achieved an R0 or R1 resection with up-front surgery or surgery after neoadjuvant chemoradiation therapy (70% vs. 71%, respectively). An R0 resection was more likely to occur after neoadjuvant therapy.[1] These observations are true even for high-grade tumors, where the ability to achieve R0 or R1 resections was the major predictor of EFS. Treatment with neoadjuvant chemoradiation therapy resulted in lower doses of radiation therapy and achieved greater rates of R0 resections.[3] Resectability should be determined at the time of diagnosis. While there should be an emphasis on achieving negative margins without loss of form or function, given the variability of chemosensitivity of such diverse tumors, it may be better to tailor the resection to histology for each patient.

If the initial operation fails to achieve pathologically negative tissue margins or if the initial surgery was done without the knowledge that cancer was present, a re-excision of the affected area is performed to obtain clear, but not necessarily wide, margins.[4-7] This surgical tenet is true even if no mass is detected by magnetic resonance imaging after initial surgery.[8]; [9][Level of evidence C1]

Regional lymph node metastases at diagnosis are unusual and are most often seen in patients with epithelioid and clear cell sarcomas.[10,11] Sentinel lymph node biopsy as a staging procedure in soft tissue sarcoma remains controversial. However, it may help manage selected cases in adults with clear cell sarcoma and epithelioid sarcoma. There are insufficient data to support the use of sentinel lymph node biopsy in the management of pediatric patients with other NRSTS.[12-17]

### Radiation Therapy

Considerations for radiation therapy are based on the potential for surgery, with or without chemotherapy, to obtain local control without severe injury to critical organs, compromise of function, or significant cosmetic or psychological impairment. This will vary according to the following:

- Patient variables (e.g., age and sex).
- Tumor variables (e.g., histopathology, site, size, and grade).
- Surgery and subsequent margin status.
- Expectations for radiation-induced morbidities (e.g., impaired bone or muscle development, organ damage, or subsequent neoplasms).

Radiation therapy can be given preoperatively or postoperatively. It can also be used as definitive therapy in rare situations in which surgical resection is not performed.[18] Radiation field size and dose will be based on patient and tumor variables and the surgical procedure.[19] Radiation therapy is associated with improved OS compared with surgery alone when delivered preoperatively or postoperatively.[20]

Brachytherapy and intraoperative radiation may be applicable in select situations.[21-23]; [24][Level of evidence C2]

#### Preoperative radiation therapy

Preoperative radiation therapy has been associated with excellent local control rates.[25-27] The advantages of this approach include treating smaller tissue volumes without the need to treat a postsurgical bed and somewhat lower radiation doses because relative hypoxia from surgical disruption of vasculature and scarring is not present. Preoperative radiation therapy has been associated with an increased rate of wound complications in adults, primarily in lower extremity tumors. However, the degree of these complications is questionable.[28] Conversely, preoperative radiation therapy may lead to less fibrosis than with postoperative approaches, perhaps because of the smaller treatment volume and dose.[29] Radiation techniques, like proton-beam radiation therapy can facilitate normal tissue sparing. Compared with 3-dimensional conformal radiation therapy, intensity-modulated radiation therapy may decrease radiation dose to the skin and epiphysis when irradiating extremity sarcomas, which can translate into decreased fibrosis or growth impairment.[30,31]

#### Postoperative radiation therapy

Radiation therapy can also be given postoperatively. In general, radiation is indicated for patients with inadequate surgical margins and for larger, high-grade tumors.[32,33] This is particularly important in high-grade tumors with tumor margins smaller than 1 cm.[34,35]; [36][Level of evidence C3] With combined R0 (negative margin) surgery and radiation therapy, local control of the primary tumor can be achieved in about 90% of patients with extremity sarcomas, 70% to 75% of patients with retroperitoneal sarcomas, and 80% of patients overall.[21,37-40]

Retroperitoneal sarcomas are unique in that the radiosensitivity of the bowel increases the risk of injury and makes postoperative radiation therapy less desirable.[41,42] Postoperative adhesions and bowel immobility can increase the risk of damage from any given radiation dose. This contrasts with the preoperative approach in which the tumor often displaces bowel outside of the radiation field, and any exposed bowel is more mobile, which decreases exposure to specific bowel segments.

#### Dose and volume

Radiation volume and dose depend on the patient, tumor, and surgical variables noted above, as well as the following:

- Patient age and growth potential.
- Ability to avoid critical organs, epiphyseal plates, and lymphatics (but not the neurovascular bundles that are relatively radiation tolerant).
- Functional/cosmetic outcome.

Radiation doses are typically 45 Gy to 50 Gy preoperatively, and as high as 60 Gy to very small volumes at highest risk when postoperative resection margins are predicted to be microscopically or grossly positive. Planned brachytherapy is an option if the resection is predicted to be subtotal. This can be accomplished with a simultaneously integrated boost dose (i.e., higher dose area within the larger lower dose volume) or administered with a small field of radiation after the initial volume is treated with a dose of 45 Gy to 50 Gy. However, data documenting the efficacy of a postoperative boost to areas with microscopically positive margins are lacking.[43] The postoperative radiation dose is 55 Gy to 60 Gy for R0 resections, up to 65 Gy for R1 resections (microscopic positive margins), and higher when unresectable gross residual disease exists, depending on overall treatment goals (e.g., definitive local control vs. palliation).

The COG analyzed local recurrence (LR) for NRSTS after radiation therapy in patients treated in the ARST0332 trial.[3] Patients younger than 30 years with high-grade NRSTS received radiation therapy (55.8 Gy) for an R1, 5 cm or smaller tumor (arm B); radiation therapy (55.8 Gy) with chemotherapy for an R0/R1, larger than 5 cm tumor (arm C); or neoadjuvant radiation therapy (45 Gy) with chemotherapy plus delayed surgery, chemotherapy, and postoperative boost to 10.8 Gy for an R0, smaller than 5 mm margins tumor or R1 tumor, or 19.8 Gy for R2 or unresected tumors (arm D).

- Of 193 eligible patients, 24 had local recurrences (arm B: 1 of 15 [6.7%], arm C: 7 of 65 [10.8%], arm D: 16 of 113 [14.2%]) with a median time to local recurrence of 1.1 years (range, 0.11–5.27 years).
- Of 95 patients eligible for delayed surgery after neoadjuvant therapy, 89 (93.7%) achieved R0/R1 margins.
- Overall local control after radiation therapy were as follows: R0, 106 of 109 (97%); R1, 51 of 60 (85%); and R2/unresectable, 2 of 6 (33%).
- The authors concluded that risk-based treatment for young patients with high-grade NRSTS treated on ARST0332 produced very high local control, particularly after R0 resection (97%), despite lower-than-standard radiation therapy doses.

Radiation margins are typically 2 cm to 4 cm longitudinally and encompass fascial planes axially.[44,45]

Radiation therapy was used in the COG ARST1321 (https://www.cancer.gov/clinicaltrials/NCT02180867) trial.

### Chemotherapy

The role of postoperative chemotherapy remains unclear.[46]

Evidence (lack of clarity regarding postoperative chemotherapy):

1. A meta-analysis of data from all randomized trials of adults with soft tissue sarcoma observed the following:[47]
  - Recurrence-free survival was better with postoperative chemotherapy for patients with high-grade tumors larger than 5 cm.
2. In a European trial, adults with completely resected soft tissue sarcoma were randomly assigned to observation or postoperative chemotherapy with ifosfamide and doxorubicin.[48][Level of evidence A1]
  - Postoperative chemotherapy was not associated with improved EFS or OS.
  - It is difficult to extrapolate this trial to pediatric patients because the trial included: (1) a wide variety of histologies; (2) a relatively low dose of ifosfamide; (3) patients assigned to chemotherapy had definitive radiation delayed until completion of chemotherapy; and (4) almost one-half of the patients in the trial had intermediate-grade tumors.
  - In the discussion section, the authors merged their patients with previously published series, including those from the European meta-analysis, and concluded that the results suggested a benefit for postoperative chemotherapy.
3. The largest prospective pediatric trial failed to demonstrate any benefit with postoperative vincristine, dactinomycin, cyclophosphamide, and doxorubicin.[37]
4. Doxorubicin and ifosfamide were used in the risk-based COG ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) trial.[1][Level of evidence C1]
  - Although this was not a randomized study, results at 2.6 years showed that patients with high-risk (>5 cm and high grade), grossly resected, nonmetastatic tumors who were treated with radiation therapy and postoperative doxorubicin and ifosfamide had a 5-year EFS rate of 67.2% and an OS rate of 78%. However, this study did not have a comparison group of patients who did not receive chemotherapy.
  - In patients with metastatic disease treated with preoperative chemotherapy and radiation therapy, the estimated 5-year EFS rate was 21.2%, and the OS rate was 35.5%.

### Targeted Therapy

The use of angiogenesis and mammalian target of rapamycin (mTOR) inhibitors has been explored in the treatment of adult patients with soft tissue sarcomas but not in pediatric patients. Other targeted therapy agents are reported for specific tumor types in the following sections.

Evidence (targeted therapy in adults with soft tissue sarcoma):

1. In a trial of 711 adult patients who achieved a response or stable disease after chemotherapy, patients were randomly assigned to receive ridaforolimus (a rapamycin inhibitor) or placebo.[49]
  - The administration of ridaforolimus was associated with a 3-week improvement in progression-free survival (PFS) when compared with placebo.
2. In another trial of 371 randomly assigned adult patients with metastatic soft tissue sarcoma that progressed after chemotherapy, pazopanib (a multitargeted receptor tyrosine kinase inhibitor) was compared with placebo.[50]
  - The median PFS for the pazopanib arm was 4.6 months, compared with 1.6 months for the placebo arm. OS was not different between the two arms.
3. In a study of 182 previously treated adult patients with recurrent liposarcoma, leiomyosarcoma, synovial sarcoma, and other sarcomas, patients were randomly assigned to receive either regorafenib or placebo.[51]
  - Patients with nonadipocytic tumors who were treated with regorafenib had significant improvements in PFS when compared with patients who were treated with placebo.
4. The COG and NRG Oncology cancer consortia conducted a randomized trial of pazopanib added to neoadjuvant chemotherapy (doxorubicin and ifosfamide) and preoperative radiation therapy in pediatric (older than 2 years) and adult patients with NRSTS. Patients with intermediate- or high-grade disease whose tumors were larger than 5 cm were eligible. The end point of the trial was pathological tumor response after adjuvant therapy. Study entry was closed early because the planned interim analysis showed that the pathological response boundary was crossed. Eighty-one patients were enrolled, but only 42 (52%) were available for response data (17 patients from each group discontinued therapy for either progression, unacceptable toxicity, or patient or physician choice).[52,53]
  - Four of 18 patients (22%) in the control group had greater than 90% necrosis at resection, compared with 14 of 24 patients (58%) in the group treated with pazopanib, meeting the criteria for early stopping of the study.
  - Toxicity was greater in the pazopanib group, mainly resulting from increased myelosuppression. Wound complications were also more frequent in the pazopanib group.
  - With longer follow-up, the investigators were able to analyze the secondary objectives of OS and EFS.[54] At a median follow-up of 3.3 years (range, 0.1–5.8 years), the 3-year EFS rate for all patients in the intent-to-treat analysis was 52.5% for patients who received pazopanib and 50.6% for those who did not (log-rank P = .8677). The 3-year OS rate was 75.7% for patients who received pazopanib and 65.4% for the control group (log-rank P = .1919). However, the study was not powered to evaluate these end points.

### References

Spunt SL, Million L, Chi YY, et al.: A risk-based treatment strategy for non-rhabdomyosarcoma soft-tissue sarcomas in patients younger than 30 years (ARST0332): a Children's Oncology Group prospective study. Lancet Oncol 21 (1): 145-161, 2020.31786124
Douglass DP, Coffin CM, Randall RL, et al.: Clinical features and outcomes of young patients with low-grade non-rhabdomyosarcoma soft tissue sarcomas treated with a risk-based strategy: A report from Children's Oncology Group study ARST0332. Pediatr Blood Cancer 71 (8): e31062, 2024.38757485
Million L, Hayes-Jordan A, Chi YY, et al.: Local Control For High-Grade Nonrhabdomyosarcoma Soft Tissue Sarcoma Assigned to Radiation Therapy on ARST0332: A Report From the Childrens Oncology Group. Int J Radiat Oncol Biol Phys 110 (3): 821-830, 2021.33548339
Sugiura H, Takahashi M, Katagiri H, et al.: Additional wide resection of malignant soft tissue tumors. Clin Orthop (394): 201-10, 2002.11795735 21654045
Cecchetto G, Guglielmi M, Inserra A, et al.: Primary re-excision: the Italian experience in patients with localized soft-tissue sarcomas. Pediatr Surg Int 17 (7): 532-4, 2001.11666052 21522149
Chui CH, Spunt SL, Liu T, et al.: Is reexcision in pediatric nonrhabdomyosarcoma soft tissue sarcoma necessary after an initial unplanned resection? J Pediatr Surg 37 (10): 1424-9, 2002.12378447
Paulino AC, Ritchie J, Wen BC: The value of postoperative radiotherapy in childhood nonrhabdomyosarcoma soft tissue sarcoma. Pediatr Blood Cancer 43 (5): 587-93, 2004.15382277
Kaste SC, Hill A, Conley L, et al.: Magnetic resonance imaging after incomplete resection of soft tissue sarcoma. Clin Orthop (397): 204-11, 2002.11953612 21950173
Chandrasekar CR, Wafa H, Grimer RJ, et al.: The effect of an unplanned excision of a soft-tissue sarcoma on prognosis. J Bone Joint Surg Br 90 (2): 203-8, 2008.18256089
Daigeler A, Kuhnen C, Moritz R, et al.: Lymph node metastases in soft tissue sarcomas: a single center analysis of 1,597 patients. Langenbecks Arch Surg 394 (2): 321-9, 2009.18594854
Mazeron JJ, Suit HD: Lymph nodes as sites of metastases from sarcomas of soft tissue. Cancer 60 (8): 1800-8, 1987.3308055
Neville HL, Andrassy RJ, Lally KP, et al.: Lymphatic mapping with sentinel node biopsy in pediatric patients. J Pediatr Surg 35 (6): 961-4, 2000.10873044 20329445
Neville HL, Raney RB, Andrassy RJ, et al.: Multidisciplinary management of pediatric soft-tissue sarcoma. Oncology (Huntingt) 14 (10): 1471-81; discussion 1482-6, 1489-90, 2000.11098512 20549994
Kayton ML, Delgado R, Busam K, et al.: Experience with 31 sentinel lymph node biopsies for sarcomas and carcinomas in pediatric patients. Cancer 112 (9): 2052-9, 2008.18338809
Dall'Igna P, De Corti F, Alaggio R, et al.: Sentinel node biopsy in pediatric patients: the experience in a single institution. Eur J Pediatr Surg 24 (6): 482-7, 2014.25478665
Parida L, Morrisson GT, Shammas A, et al.: Role of lymphoscintigraphy and sentinel lymph node biopsy in the management of pediatric melanoma and sarcoma. Pediatr Surg Int 28 (6): 571-8, 2012.22526545
Alcorn KM, Deans KJ, Congeni A, et al.: Sentinel lymph node biopsy in pediatric soft tissue sarcoma patients: utility and concordance with imaging. J Pediatr Surg 48 (9): 1903-6, 2013.24074665
Haas RL, Gronchi A, van de Sande MAJ, et al.: Perioperative Management of Extremity Soft Tissue Sarcomas. J Clin Oncol 36 (2): 118-124, 2018.29220299
Crompton JG, Ogura K, Bernthal NM, et al.: Local Control of Soft Tissue and Bone Sarcomas. J Clin Oncol 36 (2): 111-117, 2018.29220297
Nussbaum DP, Rushing CN, Lane WO, et al.: Preoperative or postoperative radiotherapy versus surgery alone for retroperitoneal sarcoma: a case-control, propensity score-matched analysis of a nationwide clinical oncology database. Lancet Oncol 17 (7): 966-975, 2016.27210906
Merchant TE, Parsh N, del Valle PL, et al.: Brachytherapy for pediatric soft-tissue sarcoma. Int J Radiat Oncol Biol Phys 46 (2): 427-32, 2000.10661350 20124966
Schomberg PJ, Gunderson LL, Moir CR, et al.: Intraoperative electron irradiation in the management of pediatric malignancies. Cancer 79 (11): 2251-6, 1997.9179074 97322584
Nag S, Shasha D, Janjan N, et al.: The American Brachytherapy Society recommendations for brachytherapy of soft tissue sarcomas. Int J Radiat Oncol Biol Phys 49 (4): 1033-43, 2001.11240245 21135728
Viani GA, Novaes PE, Jacinto AA, et al.: High-dose-rate brachytherapy for soft tissue sarcoma in children: a single institution experience. Radiat Oncol 3: 9, 2008.18423047
Virkus WW, Mollabashy A, Reith JD, et al.: Preoperative radiotherapy in the treatment of soft tissue sarcomas. Clin Orthop (397): 177-89, 2002.11953609 21950170
Zagars GK, Ballo MT, Pisters PW, et al.: Preoperative vs. postoperative radiation therapy for soft tissue sarcoma: a retrospective comparative evaluation of disease outcome. Int J Radiat Oncol Biol Phys 56 (2): 482-8, 2003.12738324
Dickie C, Parent A, Griffin AM, et al.: The value of adaptive preoperative radiotherapy in management of soft tissue sarcoma. Radiother Oncol 122 (3): 458-463, 2017.28169043
O'Sullivan B, Davis AM, Turcotte R, et al.: Preoperative versus postoperative radiotherapy in soft-tissue sarcoma of the limbs: a randomised trial. Lancet 359 (9325): 2235-41, 2002.12103287 22100115
Davis AM, O'Sullivan B, Turcotte R, et al.: Late radiation morbidity following randomization to preoperative versus postoperative radiotherapy in extremity soft tissue sarcoma. Radiother Oncol 75 (1): 48-53, 2005.15948265
Rao AD, Chen Q, Million L, et al.: Preoperative Intensity Modulated Radiation Therapy Compared to Three-Dimensional Conformal Radiation Therapy for High-Grade Extremity Sarcomas in Children: Analysis of the Children's Oncology Group Study ARST0332. Int J Radiat Oncol Biol Phys 103 (1): 38-44, 2019.30213752
Seddon B, Grange FL, Simões R, et al.: The IMRiS Trial: A Phase 2 Study of Intensity Modulated Radiation Therapy in Extremity Soft Tissue Sarcoma. Int J Radiat Oncol Biol Phys 120 (4): 978-989, 2024.38866214
Marcus KC, Grier HE, Shamberger RC, et al.: Childhood soft tissue sarcoma: a 20-year experience. J Pediatr 131 (4): 603-7, 1997.9386667 98047898
Delaney TF, Kepka L, Goldberg SI, et al.: Radiation therapy for control of soft-tissue sarcomas resected with positive margins. Int J Radiat Oncol Biol Phys 67 (5): 1460-9, 2007.17394945
Blakely ML, Spurbeck WW, Pappo AS, et al.: The impact of margin of resection on outcome in pediatric nonrhabdomyosarcoma soft tissue sarcoma. J Pediatr Surg 34 (5): 672-5, 1999.10359161 99285656
Skytting B: Synovial sarcoma. A Scandinavian Sarcoma Group project. Acta Orthop Scand Suppl 291: 1-28, 2000.10862210 20319564
Hua C, Gray JM, Merchant TE, et al.: Treatment planning and delivery of external beam radiotherapy for pediatric sarcoma: the St. Jude Children's Research Hospital experience. Int J Radiat Oncol Biol Phys 70 (5): 1598-606, 2008.18234441
Pratt CB, Pappo AS, Gieser P, et al.: Role of adjuvant chemotherapy in the treatment of surgically resected pediatric nonrhabdomyosarcomatous soft tissue sarcomas: A Pediatric Oncology Group Study. J Clin Oncol 17 (4): 1219, 1999.10561182 20029911
Karakousis CP, Driscoll DL: Treatment and local control of primary extremity soft tissue sarcomas. J Surg Oncol 71 (3): 155-61, 1999.10404131
Zagars GK, Ballo MT, Pisters PW, et al.: Prognostic factors for disease-specific survival after first relapse of soft-tissue sarcoma: analysis of 402 patients with disease relapse after initial conservative surgery and radiotherapy. Int J Radiat Oncol Biol Phys 57 (3): 739-47, 2003.14529779
Raut CP, Miceli R, Strauss DC, et al.: External validation of a multi-institutional retroperitoneal sarcoma nomogram. Cancer 122 (9): 1417-24, 2016.26916507
Baldini EH, Wang D, Haas RL, et al.: Treatment Guidelines for Preoperative Radiation Therapy for Retroperitoneal Sarcoma: Preliminary Consensus of an International Expert Panel. Int J Radiat Oncol Biol Phys 92 (3): 602-12, 2015.26068493
Bishop AJ, Zagars GK, Torres KE, et al.: Combined Modality Management of Retroperitoneal Sarcomas: A Single-Institution Series of 121 Patients. Int J Radiat Oncol Biol Phys 93 (1): 158-65, 2015.26130233
Al Yami A, Griffin AM, Ferguson PC, et al.: Positive surgical margins in soft tissue sarcoma treated with preoperative radiation: is a postoperative boost necessary? Int J Radiat Oncol Biol Phys 77 (4): 1191-7, 2010.20056340
Wang D, Bosch W, Kirsch DG, et al.: Variation in the gross tumor volume and clinical target volume for preoperative radiotherapy of primary large high-grade soft tissue sarcoma of the extremity among RTOG sarcoma radiation oncologists. Int J Radiat Oncol Biol Phys 81 (5): e775-80, 2011.21277104
Bahig H, Roberge D, Bosch W, et al.: Agreement among RTOG sarcoma radiation oncologists in contouring suspicious peritumoral edema for preoperative radiation therapy of soft tissue sarcoma of the extremity. Int J Radiat Oncol Biol Phys 86 (2): 298-303, 2013.23474110
Ferrari A: Role of chemotherapy in pediatric nonrhabdomyosarcoma soft-tissue sarcomas. Expert Rev Anticancer Ther 8 (6): 929-38, 2008.18533802
Adjuvant chemotherapy for localised resectable soft-tissue sarcoma of adults: meta-analysis of individual data. Sarcoma Meta-analysis Collaboration. Lancet 350 (9092): 1647-54, 1997.9400508 98063155
Woll PJ, Reichardt P, Le Cesne A, et al.: Adjuvant chemotherapy with doxorubicin, ifosfamide, and lenograstim for resected soft-tissue sarcoma (EORTC 62931): a multicentre randomised controlled trial. Lancet Oncol 13 (10): 1045-54, 2012.22954508
Demetri GD, Chawla SP, Ray-Coquard I, et al.: Results of an international randomized phase III trial of the mammalian target of rapamycin inhibitor ridaforolimus versus placebo to control metastatic sarcomas in patients after benefit from prior chemotherapy. J Clin Oncol 31 (19): 2485-92, 2013.23715582
van der Graaf WT, Blay JY, Chawla SP, et al.: Pazopanib for metastatic soft-tissue sarcoma (PALETTE): a randomised, double-blind, placebo-controlled phase 3 trial. Lancet 379 (9829): 1879-86, 2012.22595799
Mir O, Brodowicz T, Italiano A, et al.: Safety and efficacy of regorafenib in patients with advanced soft tissue sarcoma (REGOSARC): a randomised, double-blind, placebo-controlled, phase 2 trial. Lancet Oncol 17 (12): 1732-1742, 2016.27751846
Weiss AR, Chen YL, Scharschmidt TJ, et al.: Pathological response in children and adults with large unresected intermediate-grade or high-grade soft tissue sarcoma receiving preoperative chemoradiotherapy with or without pazopanib (ARST1321): a multicentre, randomised, open-label, phase 2 trial. Lancet Oncol 21 (8): 1110-1122, 2020.32702309
Kayton ML, Weiss AR, Xue W, et al.: Neoadjuvant pazopanib in nonrhabdomyosarcoma soft tissue sarcomas (ARST1321): A report of major wound complications from the Children's Oncology Group and NRG Oncology. J Surg Oncol 127 (5): 871-881, 2023.36779385
Weiss AR, Chen YL, Scharschmidt TJ, et al.: Outcomes After Preoperative Chemoradiation With or Without Pazopanib in Non-Rhabdomyosarcoma Soft Tissue Sarcoma: A Report From Children's Oncology Group and NRG Oncology. J Clin Oncol 41 (31): 4842-4848, 2023.37523624

## Special Considerations for the Treatment of Children With Soft Tissue Sarcoma

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Multidisciplinary evaluation in pediatric cancer centers that have surgical and radiotherapeutic expertise is of critical importance to ensure the best clinical outcome for these patients. Although surgery with or without radiation therapy can be curative for a significant proportion of patients, the addition of chemotherapy might benefit subsets of children with the disease. Therefore, enrollment in clinical trials is encouraged. Clinical trials for children and adolescents with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Many therapeutic strategies for children and adolescents with soft tissue tumors are similar to those for adult patients, although there are important differences. For example, the biology of the neoplasm in pediatric patients may differ dramatically from that of the adult lesion. Additionally, limb-sparing procedures are more difficult to perform in pediatric patients. The morbidity associated with radiation therapy, particularly in infants and young children, may be much greater than that observed in adults.[3]

Improved outcomes with multimodality therapy in adults and children with soft tissue sarcomas over the past 20 years have caused increasing concern about the potential long-term side effects of this therapy in children. To maximize tumor control and minimize long-term morbidity, treatment must be individualized for children and adolescents with nonrhabdomyosarcomatous soft tissue sarcoma. These patients should be enrolled in prospective studies that accurately assess any potential complications.[4]

### References

Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Suit H, Spiro I: Radiation as a therapeutic modality in sarcomas of the soft tissue. Hematol Oncol Clin North Am 9 (4): 733-46, 1995.7490238 96015091
Hawkins DS, Black JO, Orbach D, et al.: Nonrhabdomyosarcoma soft-tissue sarcomas. In: Blaney SM, Helman LJ, Adamson PC, eds.: Pizzo and Poplack's Pediatric Oncology. 8th ed. Wolters Kluwer, 2020, pp 721-46.

## Treatment of Adipocytic Tumors

Adipocytic tumors account for less than 10% of soft tissue lesions in patients younger than 20 years. The most common adipocytic tumors in children are lipomas and lipoblastomas.

Table 11 summarizes the adipocytic neoplasms seen in pediatric patients and includes information about their corresponding clinico-pathological and molecular features.[1]

Table 11. Adipocytic Neoplasms in Pediatric Population^a^

Adipocytic Tumors | Frequency [2,3] | Epidemiology | Predilection Site(s) | Histology | Cytogenetic/Molecular Alterations
Benign
Lipoma | 64%–70% (including variants) | • Solitary: M = F | Trunk. | Monotonous sheets of mature adipocytes. | Chromosomes 12q (HMGA2), 13q and 6p.
Lipoma | 64%–70% (including variants) | • Multiple: M > F | Trunk. | Monotonous sheets of mature adipocytes. | Chromosomes 12q (HMGA2), 13q and 6p.
Lipoma | 64%–70% (including variants) | • Uncommon in the first 2 decades of life. | Trunk. | Monotonous sheets of mature adipocytes. | Chromosomes 12q (HMGA2), 13q and 6p.
Lipoma | 64%–70% (including variants) | • Most common between age 40–60 years. | Trunk. | Monotonous sheets of mature adipocytes. | Chromosomes 12q (HMGA2), 13q and 6p.
Angiolipoma | 4%–28% | • M > F | Trunk and extremities. | • Mature adipocytic proliferation. | —
Angiolipoma | 4%–28% | • Most common in late teens or early twenties. | Trunk and extremities. | • Vascular proliferation (capillary proliferation with fibrin thrombi). | —
Lipoblastoma | 18%–30% | • M > F | Trunk and extremities. | • Lobular architecture. | Chromosome 8q (PLAG1) rearrangement.
Lipoblastoma | 18%–30% | • M > F | Trunk and extremities. | • Zones of maturation. | Chromosome 8q (PLAG1) rearrangement.
Lipoblastoma | 18%–30% | • <3 years old (90%) | Trunk and extremities. | • Primitive stellate cells. | Chromosome 8q (PLAG1) rearrangement.
Lipoblastoma | 18%–30% | • <3 years old (90%) | Trunk and extremities. | • Multivacuolated lipoblasts. | Chromosome 8q (PLAG1) rearrangement.
Lipoblastoma | 18%–30% | • <3 years old (90%) | Trunk and extremities. | • Myxoid area with prominent plexiform vessels. | Chromosome 8q (PLAG1) rearrangement.
Hibernoma | 2% | • M = F | Back (scapular area), chest wall, axilla and inguinal regions. | • Lobular architecture. | Chromosome 11q13-21 rearrangement.
Hibernoma | 2% | • Rare in the first 2 decades of life (5%). | Back (scapular area), chest wall, axilla and inguinal regions. | • Different types of cells: brown fat cells, multivacuolated lipoblasts, mature fat cells. | Chromosome 11q13-21 rearrangement.
Hibernoma | 2% | • 60% occur in the 3rd and 4th decades of life. | Back (scapular area), chest wall, axilla and inguinal regions. | • Prominent capillary network (less pronounced than lipoblastoma and myxoid liposarcoma). | Chromosome 11q13-21 rearrangement.
Intermediate
Atypical lipomatous tumor/well-differentiated liposarcoma | Rare | • M = F | Extremities, head and neck, trunk. | • Mature adipocytic proliferation. | Supernumerary ring and giant marker chromosome 12q14-15 (MDM2).
Atypical lipomatous tumor/well-differentiated liposarcoma | Rare | • Extremely rare in children (associated with Li-Fraumeni syndrome). | Extremities, head and neck, trunk. | • Significant variation in size. | Supernumerary ring and giant marker chromosome 12q14-15 (MDM2).
Atypical lipomatous tumor/well-differentiated liposarcoma | Rare | • Peak incidence is 6th decade of life. | Extremities, head and neck, trunk. | • Hyperchromatic nuclei with atypia. | Supernumerary ring and giant marker chromosome 12q14-15 (MDM2).
Malignant
Myxoid liposarcoma | 4% | • F > M | Extremities, trunk, head and neck and abdominal regions. | • Nodular architecture. | Recurrent t(12;16)(q13;p11) resulting in FUS::DDIT3 gene fusion.
Myxoid liposarcoma | 4% | • F > M | Extremities, trunk, head and neck and abdominal regions. | • Mixture of round to spindle nonlipogenic cells and lipoblasts. | Recurrent t(12;16)(q13;p11) resulting in FUS::DDIT3 gene fusion.
Myxoid liposarcoma | 4% | • The most common liposarcoma in children (2nd decade of life), but less frequent than adults. | Extremities, trunk, head and neck and abdominal regions. | • Prominent myxoid stroma with chicken-wire vasculature. | Recurrent t(12;16)(q13;p11) resulting in FUS::DDIT3 gene fusion.
Myxoid liposarcoma | 4% | • The most common liposarcoma in children (2nd decade of life), but less frequent than adults. | Extremities, trunk, head and neck and abdominal regions. | • Variants seen in children: pleomorphic and spindle cell subtypes. | Recurrent t(12;16)(q13;p11) resulting in FUS::DDIT3 gene fusion.
Myxoid liposarcoma | 4% | • Peak incidence is 4th and 5th decades of life. | Extremities, trunk, head and neck and abdominal regions. | • Progression to round cell morphology is uncommon in children. | Recurrent t(12;16)(q13;p11) resulting in FUS::DDIT3 gene fusion.
Dedifferentiated liposarcoma | Rare | • Reported in an 8-year old with a well-differentiated liposarcoma.[4] | • Lower extremity in a single case report of pediatric patient.[4] | • Transition from a well-differentiated liposarcoma to nonlipogenic, high-grade sarcoma. | Supernumerary ring and giant marker chromosome 12q14-15 (MDM2).
Dedifferentiated liposarcoma | Rare | • Dedifferentiation occurs in up to 10% of well-differentiated liposarcomas in adults. | • Retroperitoneum (adults). | • Heterologous differentiation (5%–10%). | Supernumerary ring and giant marker chromosome 12q14-15 (MDM2).
Dedifferentiated liposarcoma | Rare | • Peak incidence is 6th decade of life. | • Retroperitoneum (adults). | • Heterologous differentiation (5%–10%). | Supernumerary ring and giant marker chromosome 12q14-15 (MDM2).
Pleomorphic liposarcoma | Rare/not reported | • Peak incidence of pleomorphic liposarcoma is 7th decade of life. | • Extremities (adults). | • Pleomorphic lipoblasts. | —
Pleomorphic liposarcoma | Rare/not reported | • The subtype has been reported in the settings of Li-Fraumeni [5] and Muir-Torre syndromes.[6] | • Extremities (adults). | • Background of a high-grade, pleomorphic sarcoma (non-lipogenic). | —

M = male; F = female; HGMA2 = high-mobility group AT-hook 2; PLAG1 = pleomorphic adenoma gene 1; MDM2 = mouse double minute 2 homolog; FUS = fused in sarcoma; DDIT3 = DNA damage inducible transcript 3.

^a^Reprinted from Seminars in Diagnostic Pathology (https://www.sciencedirect.com/journal/seminars-in-diagnostic-pathology), Volume 36, Issue 2, Putra J, Al-Ibraheemi A, Adipocytic tumors in Children: A contemporary review, Pages 95–104, Copyright 2019, with permission from Elsevier.[1]

### Liposarcoma, Well-Differentiated, Not Otherwise Specified (NOS)

Liposarcoma is rare in the pediatric population and accounts for 3% of soft tissue sarcoma in patients younger than 20 years (see Table 1).

In a review of 182 pediatric patients with adult-type sarcomas, only 14 had a diagnosis of liposarcoma.[7] One retrospective study identified 34 patients younger than 22 years from 1960 to 2011.[8] There were roughly equal numbers of male and female patients, and the median age was 18 years. In an international clinico-pathological review, the characteristics of 82 cases of pediatric liposarcoma were reported.[9] The median age was 15.5 years, and females were more commonly affected. In both reports, most patients had myxoid liposarcoma.[8,9]

A literature review of 275 cases of pediatric liposarcoma showed that:[10]

- Myxoid liposarcoma was the most common histology (68%), followed by well-differentiated liposarcoma (10.5%).
- Twelve percent of patients died of disease, and most of the deaths occurred in patients with the pleomorphic and myxoid pleomorphic subtypes.
- About 70% of patients with myxoid and well-differentiated liposarcoma were treated with surgery only. The overall clinical outcomes for these groups of patients were excellent, with no evidence of disease in 114 of 127 patients.
- In contrast, more than 50% of patients with pleomorphic liposarcoma received radiation therapy and chemotherapy in addition to surgery, and their clinical outcome was suboptimal, with no evidence of disease in only 5 of 10 patients.
- Germline TP53 pathogenic variants were seen in two patients with myxoid pleomorphic liposarcoma and two patients with well-differentiated liposarcoma who had a family history compatible with Li-Fraumeni syndrome.

#### Clinical presentation

Most liposarcomas in the pediatric and adolescent age range are low grade and located subcutaneously. Metastasis to lymph nodes is uncommon, and most metastases are pulmonary. Tumors arising in the periphery are more likely to be low grade and myxoid. Tumors arising centrally are more likely to be high grade, pleomorphic, and present with metastasis or recur with metastasis.

#### Histopathological classification

The World Health Organization (WHO) classification for liposarcoma is as follows:[11]

1. Intermediate (locally aggressive).
  - Atypical lipomatous tumor. These tumors do not metastasize unless they undergo dedifferentiation.
2. Malignant.
  - Dedifferentiated liposarcoma.
  - Myxoid liposarcoma. Pure myxoid liposarcomas are characterized by a t(12;16)(q13;p11) translocation and can metastasize, but patients usually have an excellent outcome when they do not have a round cell component.[12] Myxoid liposarcoma is the most common subtype of liposarcoma in the pediatric population.[8,9]
  - Pleomorphic liposarcoma. This is an uncommon type of liposarcoma and primarily arises in older adults.
  - Myxoid pleomorphic liposarcoma. This rare entity occurs primarily in children, adolescents, and young adults. It commonly presents in the mediastinum and is clinically aggressive.
  - Liposarcoma, well-differentiated, NOS.

#### Genomic alterations

- Atypical lipomatous tumor. This entity is characterized by supernumerary ring and giant marker chromosomes that contain chromosomal region 12q14-q15, which includes MDM2. MDM2 amplification can be detected in virtually all cases of atypical lipomatous tumor/well-differentiated liposarcoma, with nearby genes such as CDK4 and FRS2 commonly being coamplified with MDM2.[13]
- Dedifferentiated liposarcoma. This entity, like atypical lipomatous tumor, is characterized by MDM2 amplification and the supernumerary ring and giant marker chromosomes containing the chromosomal region 12q14-q15. Dedifferentiated liposarcoma contains a high number of segmental copy number alterations, but has few gene variants.[14]
- Myxoid liposarcoma. This entity is characterized by the t(12;16)(q13;p11) translocation that produces the FUS::DDIT3 gene fusion.[14] In a small percentage of cases, EWSR1 substitutes for FUS, producing the EWSR1::DDIT3 gene fusion (t(12;22)(q13;q12)). DDIT3 (previously called CHOP and GADD153) is a stress-induced gene that has an inhibitory effect on adipogenesis.[15] Myxoid liposarcoma is the most common subtype of liposarcoma in the pediatric population. Most pediatric cases show the FUS::DDIT3 gene fusion.[8,9,16]
- Pleomorphic liposarcoma. This entity is primarily a disease of older adults and lacks either DDIT3 gene rearrangements or MDM2 amplification. Cases of pleomorphic liposarcoma typically have multiple chromosomal imbalances, including variants in TP53 and NF1 observed in some cases.[17]
- Myxoid pleomorphic liposarcoma. This entity most commonly presents in the adolescent and young adult population and lacks the DDIT3 gene rearrangement of myxoid liposarcoma and the MDM2 amplification of atypical lipomatous tumor and dedifferentiated liposarcoma.[9,16,18] Instead, myxoid pleomorphic liposarcoma presents with multiple chromosomal gains and losses. Loss of Rb expression is commonly observed, sometimes in association with loss of chromosome 13q14 where RB1 is located.[18,19] Although most cases of myxoid pleomorphic liposarcoma lack TP53 variants, a minority have TP53 variants that are associated with Li-Fraumeni syndrome in some cases.[20-22]

#### Prognosis

Higher grade or central tumors are associated with a significantly higher risk of death. In an international retrospective review, the 5-year survival rate was 42% for patients with central tumors. Seven of ten patients with pleomorphic myxoid liposarcoma died of their disease.[9] In a retrospective study of 14 patients, the 5-year survival rate was 78%. Tumor grade, histological subtype, and primary location correlated with survival.[8]

#### Treatment of liposarcoma

Treatment options for liposarcoma include the following:

1. Surgery. If the tumor is not completely removed or locally recurs, a second surgery may be performed.[23-25]
2. Chemotherapy followed by surgery.
3. Surgery and radiation therapy (evidence based on adult studies).[26,27]
4. Targeted therapy (evidence based on adult studies).[28]

##### Surgery

Surgery is the most important treatment for liposarcoma. After complete surgical resection of well-differentiated or myxoid liposarcoma, the event-free survival (EFS) and overall survival (OS) rates are roughly 90%.[29] If initial surgery is incomplete, re-excision should be performed to achieve a wide margin of resection.[23-25] Local recurrences have been seen and are controlled with a second resection of the tumor, particularly for low-grade liposarcomas.

##### Chemotherapy

Chemotherapy has been used to decrease the size of liposarcoma before surgery to facilitate complete resection, particularly in central tumors.[30,31] The role of postoperative chemotherapy for liposarcoma is poorly defined. Postoperative therapy for completely resected myxoid liposarcomas does not appear to be needed. Even with the use of postoperative chemotherapy, the survival of patients with pleomorphic liposarcomas remains poor.[32]

There are limited data to support the use of trabectedin in pediatric patients.[33] Trabectedin has produced encouraging responses in adults with advanced myxoid liposarcoma.[34] In one study, adult patients with recurrent liposarcoma and leiomyosarcoma were randomly assigned to treatment with either trabectedin or dacarbazine. Patients treated with trabectedin had a 45% reduction in disease progression.[35][Level of evidence B1]

Treatment with eribulin, a nontaxane microtubule dynamics inhibitor, significantly improved survival in adult patients with recurrent liposarcoma compared with dacarbazine. The median OS was 15.6 months for patients who received eribulin, versus 8.4 months for patients who received dacarbazine. Survival differences were more pronounced in patients with dedifferentiated and pleomorphic liposarcoma. Eribulin was effective in prolonging survival of patients with either high-grade or intermediate-grade tumors.[36][Level of evidence A1] A pediatric phase I trial of eribulin did not accrue any patients with liposarcoma.[37]

##### Surgery and radiation therapy

Radiation therapy is also considered either preoperatively or postoperatively, depending on the cosmetic/functional consequences of additional surgery and radiation therapy.[38,39]

##### Targeted therapy

In a phase II, single-arm, multicenter study, 41 adult patients with unresectable or metastatic high-grade or intermediate-grade liposarcoma were treated with pazopanib at a dose of 800 mg daily.[28][Level of evidence B4]

- The progression-free survival (PFS) rate at 12 weeks was 68.3%, which was significantly greater than the null hypothesis value of 40%.
- Forty-four percent of patients experienced tumor control. One patient had a partial response, and 17 patients had stable disease.
- At 24 weeks, 39% of the patients remained progression free. The median PFS was 4.4 months, and median OS was 12.6 months.

### References

Putra J, Al-Ibraheemi A: Adipocytic tumors in Children: A contemporary review. Semin Diagn Pathol 36 (2): 95-104, 2019.30850231
Coffin CM, Alaggio R: Adipose and myxoid tumors of childhood and adolescence. Pediatr Dev Pathol 15 (1 Suppl): 239-54, 2012.22420730
Dehner LP, Gru AA: Nonepithelial Tumors and Tumor-like Lesions of the Skin and Subcutis in Children. Pediatr Dev Pathol 21 (2): 150-207, 2018 Mar-Apr.29607758
Yozu M, Symmans P, Dray M, et al.: Muir-Torre syndrome-associated pleomorphic liposarcoma arising in a previous radiation field. Virchows Arch 462 (3): 355-60, 2013.23299928
Palit A, Inamadar AC: Circumferential skin folds in a child: a case of Michelin tire baby syndrome. Indian J Dermatol Venereol Leprol 73 (1): 49-51, 2007 Jan-Feb.17314450
Goucha S, Khaled A, Zéglaoui F, et al.: Nevus lipomatosus cutaneous superficialis: Report of eight cases. Dermatol Ther (Heidelb) 1 (2): 25-30, 2011.22984661
Ferrari A, Casanova M, Collini P, et al.: Adult-type soft tissue sarcomas in pediatric-age patients: experience at the Istituto Nazionale Tumori in Milan. J Clin Oncol 23 (18): 4021-30, 2005.15767645
Stanelle EJ, Christison-Lagay ER, Sidebotham EL, et al.: Prognostic factors and survival in pediatric and adolescent liposarcoma. Sarcoma 2012: 870910, 2012.22991488
Alaggio R, Coffin CM, Weiss SW, et al.: Liposarcomas in young patients: a study of 82 cases occurring in patients younger than 22 years of age. Am J Surg Pathol 33 (5): 645-58, 2009.19194281
Baday YI, Navai SA, Hicks MJ, et al.: Pediatric liposarcoma: A case series and literature review. Pediatr Blood Cancer 68 (12): e29327, 2021.34520106
Fletcher CDM, Bridge JA, Hogendoorn P, et al., eds.: WHO Classification of Tumours of Soft Tissue and Bone. 4th ed. IARC Press, 2013.
Sreekantaiah C, Karakousis CP, Leong SP, et al.: Cytogenetic findings in liposarcoma correlate with histopathologic subtypes. Cancer 69 (10): 2484-95, 1992.1568170
Kanojia D, Nagata Y, Garg M, et al.: Genomic landscape of liposarcoma. Oncotarget 6 (40): 42429-44, 2015.26643872
Powers MP, Wang WL, Hernandez VS, et al.: Detection of myxoid liposarcoma-associated FUS-DDIT3 rearrangement variants including a newly identified breakpoint using an optimized RT-PCR assay. Mod Pathol 23 (10): 1307-15, 2010.20581806
Han J, Murthy R, Wood B, et al.: ER stress signalling through eIF2α and CHOP, but not IRE1α, attenuates adipogenesis in mice. Diabetologia 56 (4): 911-24, 2013.23314846
Peng R, Li N, Lan T, et al.: Liposarcoma in children and young adults: a clinicopathologic and molecular study of 23 cases in one of the largest institutions of China. Virchows Arch 479 (3): 537-549, 2021.33738541
Barretina J, Taylor BS, Banerji S, et al.: Subtype-specific genomic alterations define new targets for soft-tissue sarcoma therapy. Nat Genet 42 (8): 715-21, 2010.20601955
Creytens D, Folpe AL, Koelsche C, et al.: Myxoid pleomorphic liposarcoma-a clinicopathologic, immunohistochemical, molecular genetic and epigenetic study of 12 cases, suggesting a possible relationship with conventional pleomorphic liposarcoma. Mod Pathol 34 (11): 2043-2049, 2021.34168281
Hofvander J, Jo VY, Ghanei I, et al.: Comprehensive genetic analysis of a paediatric pleomorphic myxoid liposarcoma reveals near-haploidization and loss of the RB1 gene. Histopathology 69 (1): 141-147, 2016.26647907
Sinclair TJ, Thorson CM, Alvarez E, et al.: Pleomorphic myxoid liposarcoma in an adolescent with Li-Fraumeni syndrome. Pediatr Surg Int 33 (5): 631-635, 2017.28160093
Francom CR, Leoniak SM, Lovell MA, et al.: Head and neck pleomorphic myxoid liposarcoma in a child with Li-Fraumeni syndrome. Int J Pediatr Otorhinolaryngol 123: 191-194, 2019.31129458
Zare SY, Leivo M, Fadare O: Recurrent Pleomorphic Myxoid Liposarcoma in a Patient With Li-Fraumeni Syndrome. Int J Surg Pathol 28 (2): 225-228, 2020.31559875
Sugiura H, Takahashi M, Katagiri H, et al.: Additional wide resection of malignant soft tissue tumors. Clin Orthop (394): 201-10, 2002.11795735 21654045
Cecchetto G, Guglielmi M, Inserra A, et al.: Primary re-excision: the Italian experience in patients with localized soft-tissue sarcomas. Pediatr Surg Int 17 (7): 532-4, 2001.11666052 21522149
Chui CH, Spunt SL, Liu T, et al.: Is reexcision in pediatric nonrhabdomyosarcoma soft tissue sarcoma necessary after an initial unplanned resection? J Pediatr Surg 37 (10): 1424-9, 2002.12378447
Bahig H, Roberge D, Bosch W, et al.: Agreement among RTOG sarcoma radiation oncologists in contouring suspicious peritumoral edema for preoperative radiation therapy of soft tissue sarcoma of the extremity. Int J Radiat Oncol Biol Phys 86 (2): 298-303, 2013.23474110
Baldini EH, Wang D, Haas RL, et al.: Treatment Guidelines for Preoperative Radiation Therapy for Retroperitoneal Sarcoma: Preliminary Consensus of an International Expert Panel. Int J Radiat Oncol Biol Phys 92 (3): 602-12, 2015.26068493
Samuels BL, Chawla SP, Somaiah N, et al.: Results of a prospective phase 2 study of pazopanib in patients with advanced intermediate-grade or high-grade liposarcoma. Cancer 123 (23): 4640-4647, 2017.28832986
La Quaglia MP, Spiro SA, Ghavimi F, et al.: Liposarcoma in patients younger than or equal to 22 years of age. Cancer 72 (10): 3114-9, 1993.8221578
Ferrari A, Casanova M, Spreafico F, et al.: Childhood liposarcoma: a single-institutional twenty-year experience. Pediatr Hematol Oncol 16 (5): 415-21, 1999 Sep-Oct.10505317
Cecchetto G, Alaggio R, Dall'Igna P, et al.: Localized unresectable non-rhabdo soft tissue sarcomas of the extremities in pediatric age: results from the Italian studies. Cancer 104 (9): 2006-12, 2005.16161038
Huh WW, Yuen C, Munsell M, et al.: Liposarcoma in children and young adults: a multi-institutional experience. Pediatr Blood Cancer 57 (7): 1142-6, 2011.21394894
Baruchel S, Pappo A, Krailo M, et al.: A phase 2 trial of trabectedin in children with recurrent rhabdomyosarcoma, Ewing sarcoma and non-rhabdomyosarcoma soft tissue sarcomas: a report from the Children's Oncology Group. Eur J Cancer 48 (4): 579-85, 2012.22088484
Gronchi A, Bui BN, Bonvalot S, et al.: Phase II clinical trial of neoadjuvant trabectedin in patients with advanced localized myxoid liposarcoma. Ann Oncol 23 (3): 771-6, 2012.21642514
Demetri GD, von Mehren M, Jones RL, et al.: Efficacy and Safety of Trabectedin or Dacarbazine for Metastatic Liposarcoma or Leiomyosarcoma After Failure of Conventional Chemotherapy: Results of a Phase III Randomized Multicenter Clinical Trial. J Clin Oncol 34 (8): 786-93, 2016.26371143
Demetri GD, Schöffski P, Grignani G, et al.: Activity of Eribulin in Patients With Advanced Liposarcoma Demonstrated in a Subgroup Analysis From a Randomized Phase III Study of Eribulin Versus Dacarbazine. J Clin Oncol 35 (30): 3433-3439, 2017.28854066
Schafer ES, Rau RE, Berg S, et al.: A phase 1 study of eribulin mesylate (E7389), a novel microtubule-targeting chemotherapeutic agent, in children with refractory or recurrent solid tumors: A Children's Oncology Group Phase 1 Consortium study (ADVL1314). Pediatr Blood Cancer 65 (8): e27066, 2018.29719113
Lee ATJ, Thway K, Huang PH, et al.: Clinical and Molecular Spectrum of Liposarcoma. J Clin Oncol 36 (2): 151-159, 2018.29220294
Beane JD, Yang JC, White D, et al.: Efficacy of adjuvant radiation therapy in the treatment of soft tissue sarcoma of the extremity: 20-year follow-up of a randomized prospective trial. Ann Surg Oncol 21 (8): 2484-9, 2014.24756814

## Treatment of Chondro-osseous Tumors

Chondro-osseous tumors have several subtypes, including the following:

- Extraskeletal mesenchymal chondrosarcoma.
- Osteosarcoma, extraskeletal.

### Extraskeletal Mesenchymal Chondrosarcoma

Osseous and chondromatous neoplasms account for 0.8% of soft tissue sarcomas in patients younger than 20 years (see Table 1). Mesenchymal chondrosarcoma is more common in the head and neck region.

#### Histopathological features and genomic alterations

Mesenchymal chondrosarcoma is a rare tumor characterized by small round cells and hyaline cartilage, and it more commonly affects young adults.

Mesenchymal chondrosarcoma has been associated with a consistent chromosomal rearrangement. A retrospective analysis of cases of mesenchymal chondrosarcoma identified a HEY1::NCOA2 gene fusion in 10 of 15 tested specimens.[1] This gene fusion was not associated with chromosomal changes that could be detected by karyotyping. In one instance, translocation t(1;5)(q42;q32) was identified in a case of mesenchymal chondrosarcoma and shown to be associated with a novel IRF2BP::CDX1 gene fusion.[2]

A retrospective study analyzed 13 patients with mesenchymal chondrosarcoma, all with confirmed HEY1::NCOA2 gene fusions.[3]

- The median age of presentation was 19 years.
- Five patients with mesenchymal chondrosarcomas (39%) had an intraosseous presentation (skull, maxilla, palate, and mandible), while the remaining eight cases occurred in the brain/meninges, orbit, and nasal cavity.
- Microscopically, head and neck mesenchymal chondrosarcomas were characterized by primitive round cells arranged in a distinctive nested architecture and a rich staghorn vasculature.
- A cartilaginous component of hyaline cartilage islands and/or single chondrocytes were present in 69% of cases.
- A combined immunoprofile of CD99(+)/SATB2(+)/CD34(-)/STAT6(-) was typically noted.

#### Prognostic factors and prognosis

A retrospective survey of European institutions identified 113 children and adults with mesenchymal chondrosarcoma. Factors associated with better outcomes included the following:[4][Level of evidence C1]

- Lack of metastatic disease at initial presentation.
- Clear resection margins.
- Administration of postoperative chemotherapy after resection for patients with initially localized disease.

A retrospective analysis of Surveillance, Epidemiology, and End Results (SEER) Program data from 1973 to 2011 identified 205 patients with mesenchymal chondrosarcoma; 82 patients had skeletal primary tumors, and 123 patients had extraskeletal tumors.[5] The outcomes of patients with skeletal and extraskeletal primary tumors were the same. Factors associated with outcomes included the following:

- Primary site: The 5-year overall survival (OS) rate was 50% for patients with appendicular tumors, 37% for patients with axial tumors, and 74% for patients with cranial tumors.
- Metastases and tumor size: Presence of metastatic disease and larger tumor size were independently associated with an increased risk of death.

A single-institution retrospective review identified 43 cases of mesenchymal chondrosarcoma from 1979 to 2010.[6] Thirty patients with localized disease were evaluated. The mean age at diagnosis was 33 years (range, 11–65 years).

- The 5-year OS rate was 51%, and the 10-year OS rate was 37%.
- Younger age (<30 years) and male sex were associated with poorer OS and disease-free survival (DFS).
- Patients who did not receive adjuvant radiation therapy were more likely to have a local recurrence.

#### Treatment of extraskeletal mesenchymal chondrosarcoma

Treatment options for extraskeletal mesenchymal chondrosarcoma include the following:

1. Surgery.
2. Surgery preceded or followed by radiation therapy.[7,8]
3. Chemotherapy followed by surgery and additional chemotherapy. Radiation therapy may also be given.

A review of 15 patients younger than 26 years included 11 patients with soft tissue lesions from the German Cooperative Soft Tissue Sarcoma Study Group and 4 patients with primary bone lesions from the German-Austrian-Swiss Cooperative Osteosarcoma Study Group protocols. The review suggested that complete surgical removal, or incomplete resection followed by radiation therapy, was necessary for local control.[9][Level of evidence C1]

A single-institution, retrospective review identified 12 pediatric patients with mesenchymal chondrosarcoma.[10] Eleven patients presented with localized disease, and one patient presented with pulmonary nodules. Six patients received preoperative chemotherapy. All patients received postoperative chemotherapy (most commonly ifosfamide/doxorubicin) with or without radiation therapy (median dose, 59.4 Gy).

- The NCOA2 rearrangement was documented in these patients' tumors.
- The study confirmed that surgical resection is necessary for cure.
- At a median follow-up of 4.8 years, the 5-year DFS rate was 68.2% (95% confidence interval [CI], 39.8%–96.6%), and the OS rate was 88.9% (95% CI, 66.9%–100%).

A Japanese study of patients with extraskeletal myxoid chondrosarcoma and mesenchymal chondrosarcoma randomly assigned patients to treatment with either trabectedin or best supportive care.[11] The median age of patients was 38 years (range, 21–77 years).

- The OS was higher for the patients assigned to receive trabectedin than for patients assigned to receive best supportive care.

### Osteosarcoma, Extraskeletal

Extraskeletal osteosarcoma is extremely rare in the pediatric and adolescent population. Osseous and chondromatous neoplasms account for 0.8% of soft tissue sarcomas in patients younger than 20 years (see Table 1).

#### Genomic alterations

A review of 32 adult patients with extraskeletal osteosarcomas consistently revealed several alterations.[12] Frequent genomic alterations included copy number losses in CDKN2A (70%), TP53 (56%), and RB1 (49%). Variants were identified that affected methylation/demethylation (40%), chromatin remodeling (27%), and the WNT/SHH pathways (27%). Cases with simultaneous TP53 and RB1 biallelic copy number losses were associated with worse DFS and OS.

#### Prognostic factors and prognosis

Extraskeletal osteosarcoma is associated with a high risk of local recurrence and pulmonary metastasis.[13]

A single-institution retrospective review identified 43 patients with extraskeletal osteosarcoma; 37 patients had localized disease, and 6 patients presented with metastatic disease. The median age was 55 years (range, 7–81 years). Seventy-five percent of patients received chemotherapy.[14]

- The median progression-free survival (PFS) was 21 months.
- The median OS was 50 months.
- There was a trend toward better survival for patients who received chemotherapy, and a statistically significant improvement in survival for patients who received chemotherapy that included cisplatin.

In a review of 274 patients with extraskeletal osteosarcoma, the median age at diagnosis was 57 years (range, 12–91 years).[15][Level of evidence C1]

- The 5-year DFS and OS rates were significantly better for those who received chemotherapy.
- The use of an osteosarcoma-type regimen was associated with improved response rates.

The European Musculoskeletal Oncology Society performed a retrospective analysis of 266 eligible patients with extraskeletal osteosarcoma treated between 1981 and 2014. Fifty patients (19%) presented with metastatic disease.[15]

- An analysis of the 211 patients who achieved complete remission after surgical resection of the primary tumor showed a 5-year OS rate of 51% and a DFS rate of 43%.
- There was a favorable trend for survival among patients who were treated with chemotherapy that is usually employed for patients with osseous osteosarcoma.
- In a multivariable analysis, factors associated with better prognosis included younger age (<40 years), smaller tumors, and use of chemotherapy.

An analysis of SEER Program data from 1973 to 2009 identified 256 patients (6%) with extraskeletal osteosarcoma among 4,173 patients with high-grade osteosarcoma.[16]

- Compared with skeletal osteosarcoma, patients with extraskeletal osteosarcoma were more likely to be older, female, have an axial primary tumor, and have regional lymph node involvement.
- Adverse prognostic features included presence of metastatic disease, larger tumor size, older age, and axial primary tumor site.

#### Treatment of extraskeletal osteosarcoma

Treatment options for extraskeletal osteosarcoma include the following:

1. Surgery followed by chemotherapy.[13-15]

Typical chemotherapy regimens used for osteosarcoma include some combination of cisplatin, doxorubicin, high-dose methotrexate, and ifosfamide.[13-15]

For more information about the treatment of extraosseous osteosarcoma, including chemotherapy options, see Osteosarcoma and Undifferentiated Pleomorphic Sarcoma of Bone Treatment.

### References

Wang L, Motoi T, Khanin R, et al.: Identification of a novel, recurrent HEY1-NCOA2 fusion in mesenchymal chondrosarcoma based on a genome-wide screen of exon-level expression data. Genes Chromosomes Cancer 51 (2): 127-39, 2012.22034177
Nyquist KB, Panagopoulos I, Thorsen J, et al.: Whole-transcriptome sequencing identifies novel IRF2BP2-CDX1 fusion gene brought about by translocation t(1;5)(q42;q32) in mesenchymal chondrosarcoma. PLoS One 7 (11): e49705, 2012.23185413
Xu B, Rooper LM, Dermawan JK, et al.: Mesenchymal chondrosarcoma of the head and neck with HEY1::NCOA2 fusion: A clinicopathologic and molecular study of 13 cases with emphasis on diagnostic pitfalls. Genes Chromosomes Cancer 61 (11): 670-677, 2022.35672279
Frezza AM, Cesari M, Baumhoer D, et al.: Mesenchymal chondrosarcoma: prognostic factors and outcome in 113 patients. A European Musculoskeletal Oncology Society study. Eur J Cancer 51 (3): 374-81, 2015.25529371
Schneiderman BA, Kliethermes SA, Nystrom LM: Survival in Mesenchymal Chondrosarcoma Varies Based on Age and Tumor Location: A Survival Analysis of the SEER Database. Clin Orthop Relat Res 475 (3): 799-805, 2017.26975384
Kawaguchi S, Weiss I, Lin PP, et al.: Radiation therapy is associated with fewer recurrences in mesenchymal chondrosarcoma. Clin Orthop Relat Res 472 (3): 856-64, 2014.23709273
Bahig H, Roberge D, Bosch W, et al.: Agreement among RTOG sarcoma radiation oncologists in contouring suspicious peritumoral edema for preoperative radiation therapy of soft tissue sarcoma of the extremity. Int J Radiat Oncol Biol Phys 86 (2): 298-303, 2013.23474110
Baldini EH, Wang D, Haas RL, et al.: Treatment Guidelines for Preoperative Radiation Therapy for Retroperitoneal Sarcoma: Preliminary Consensus of an International Expert Panel. Int J Radiat Oncol Biol Phys 92 (3): 602-12, 2015.26068493
Dantonello TM, Int-Veen C, Leuschner I, et al.: Mesenchymal chondrosarcoma of soft tissues and bone in children, adolescents, and young adults: experiences of the CWS and COSS study groups. Cancer 112 (11): 2424-31, 2008.18438777
Bishop MW, Somerville JM, Bahrami A, et al.: Mesenchymal Chondrosarcoma in Children and Young Adults: A Single Institution Retrospective Review. Sarcoma 2015: 608279, 2015.26146478
Morioka H, Takahashi S, Araki N, et al.: Results of sub-analysis of a phase 2 study on trabectedin treatment for extraskeletal myxoid chondrosarcoma and mesenchymal chondrosarcoma. BMC Cancer 16: 479, 2016.27418251
Jour G, Wang L, Middha S, et al.: The molecular landscape of extraskeletal osteosarcoma: A clinicopathological and molecular biomarker study. J Pathol Clin Res 2 (1): 9-20, 2016.27499911
Sordillo PP, Hajdu SI, Magill GB, et al.: Extraosseous osteogenic sarcoma. A review of 48 patients. Cancer 51 (4): 727-34, 1983.6571801
Paludo J, Fritchie K, Haddox CL, et al.: Extraskeletal Osteosarcoma: Outcomes and the Role of Chemotherapy. Am J Clin Oncol 41 (9): 832-837, 2018.28622153
Longhi A, Bielack SS, Grimer R, et al.: Extraskeletal osteosarcoma: A European Musculoskeletal Oncology Society study on 266 patients. Eur J Cancer 74: 9-16, 2017.28167373
Thampi S, Matthay KK, Boscardin WJ, et al.: Clinical Features and Outcomes Differ between Skeletal and Extraskeletal Osteosarcoma. Sarcoma 2014: 902620, 2014.25294959

## Treatment of Fibroblastic and Myofibroblastic Tumors

Fibroblastic and myofibroblastic tumors have several subtypes, including the following:

a. Intermediate (locally aggressive).
  - Desmoid-type fibromatosis (previously called desmoid tumor or aggressive fibromatoses).
b. Intermediate (rarely metastasizing).
  - Dermatofibrosarcoma protuberans not otherwise specified (NOS).
  - Inflammatory myofibroblastic tumor.
    - Epithelioid inflammatory myofibroblastic sarcoma.
  - Infantile fibrosarcoma.
c. Malignant.
  - Fibrosarcoma NOS.
  - Myxofibrosarcoma.
  - Low-grade fibromyxoid sarcoma.
  - Sclerosing epithelioid fibrosarcoma.

### Desmoid-Type Fibromatosis

Desmoid-type fibromatosis has previously been called desmoid tumor or aggressive fibromatosis.

Desmoid-type fibromatosis has an extremely low potential to metastasize. The tumors are locally infiltrating, and surgical control can be challenging because of difficulty obtaining margins of resection that contain the entire infiltrating tumor.

Desmoid-type fibromatosis has a high potential for local recurrence. These tumors also have a highly variable natural history, including well documented examples of spontaneous regression.[1,2]

#### Genomic alterations

Most desmoid tumors are sporadic, but a small proportion may occur in association with a variant in the APC gene (associated with intestinal polyps and a high incidence of colon cancer). In a study of 519 patients older than 10 years with a diagnosis of desmoid-type fibromatosis, 39 patients (7.5%, a possible underestimation) were found to have familial adenomatous polyposis (FAP).[3] The patients with FAP and desmoid-type fibromatosis were younger, more often male, and had more abdominal wall or mesenteric tumors than did patients with desmoid-type fibromatosis without FAP.

Variants in exon 3 of the CTNNB1 gene are seen in more than 80% of desmoid-type fibromatosis cases. The 45F variant in exon 3 of the CTNNB1 gene has been associated with an increased risk of disease recurrence.[4]

Currently, there are no general recommendations for genetic testing in children with desmoid-type fibromatosis. Pathological and molecular characteristics of the tumor only provide guidance for screening.

A patient should be referred to a genetic counselor if there is a family history of colon cancer, congenital hyperplasia of the retinal pigment epithelium is present,[5,6] or the desmoid-type fibromatosis occurs in the abdomen or abdominal wall.[3] If the tumor has a somatic CTNNB1 variant, screening is not necessary, because the APC gene variant has not been described in this setting. If a CTNNB1 variant is not identified, screening for the APC variant may be warranted.[7,8]

Pediatric desmoid tumors can harbor additional variants in the AKT, BRAF V600E, TP53, and RET genes.[9] For more information, see the Familial Adenomatous Polyposis (FAP) section in Genetics of Colorectal Cancer.

#### Treatment of desmoid-type fibromatosis

Evaluating the benefit of treatment interventions for desmoid-type fibromatosis has been extremely difficult, because desmoid-type fibromatosis has a highly variable natural history, with partial regressions seen in up to 20% of patients.[2] Large adult series and smaller pediatric series have reported long periods of disease stabilization and even regression without systemic therapy.[10,11]; [12][Level of evidence C2] For instance, in a large placebo-controlled trial of sorafenib in adult patients with desmoid tumors, the patients who received no therapy (observation/placebo) demonstrated a 20% partial regression rate, and 46% of the patients in the placebo group had no progression at 1 year.[2]

Treatment options for desmoid-type fibromatosis include the following:

1. Observation.
2. Chemotherapy, for unresectable or recurrent tumors.
3. Tyrosine kinase inhibitors.
4. NOTCH pathway/gamma-secretase inhibitors.
5. Nonsteroidal anti-inflammatory drugs (NSAIDS).
6. Antiestrogen treatment.
7. Surgery.
8. Radiation therapy.

##### Observation

Because of the variable natural history of desmoid tumors, as outlined above, observation is sometimes a viable option. This is particularly the case for lesions that are asymptomatic, do not pose a danger to vital organs, or are incompletely resected.[11,13-19]

A global consensus meeting that involved sarcoma experts with experience in both adult and pediatric desmoid tumor was organized to define the appropriate management of these tumors. The Desmoid Tumor Working Group suggested that an initial active surveillance approach does not influence the efficacy of subsequent treatments. They suggested that active therapy should only be considered in cases of persistent progression or symptoms. Active surveillance includes continuous monitoring with a first magnetic resonance imaging within 1 to 2 months of diagnosis, followed by scans in 3- to 6-month intervals. When the disease is located in critical structures that may pose significant morbidity, such as the mesentery and head and neck region, earlier treatment decisions should be made.[20]

Evidence (observation vs. initial surgery):

1. A nonrandomized prospective cohort study included 771 patients with desmoid-type fibromatosis who were referred for second opinion and molecular analysis from 22 referral centers in France. The study compared initial surgery with initial observation.[21][Level of evidence C2]
  - There was no difference in event-free survival (EFS) rates between the two groups (53% vs. 58%; P = .415).
  - Among patients with favorable tumor locations (defined as abdominal wall, intra-abdominal, breast, digestive viscera, and lower limb), the 2-year EFS rate was similar in patients who underwent surgery (70%) or were observed (63%; P = .41).
  - Among patients with tumors in unfavorable locations (defined as chest wall, head and neck, and upper limb), the 2-year EFS rate was significantly better for those treated nonsurgically (52%) compared with those who underwent initial surgery (25%; P = .001).
2. There were 173 patients with desmoid-type fibromatosis who were treated on European paediatric Soft Tissue Sarcoma Study Group (EpSSG) studies since 2005. Thirteen patients (8%) had biopsies only (no further treatment), 65 patients (42%) received chemotherapy only, 31 patients (20%) underwent surgery only, 36 patients (23%) had both chemotherapy and surgery, and 9 patients (6%) received radiation therapy in addition to other therapies.[22][Level of evidence C2]
  - All patients were alive at the time of analysis.
  - The authors concluded that the conservative nonsurgical approach did not compromise outcome in pediatric patients.

##### Chemotherapy, for unresectable or recurrent tumors

The following chemotherapy regimens have been used to treat desmoid-type fibromatosis:

- Methotrexate and vinblastine: This combination produced objective responses in about one-third of patients with unresectable or recurrent desmoid-type fibromatosis.[23]
- Doxorubicin and dacarbazine: A series of mainly adult patients with FAP and unresectable desmoid-type fibromatosis that were unresponsive to hormone therapy showed that doxorubicin plus dacarbazine followed by meloxicam (an NSAID) can be safely administered and can induce responses.[24]
- Pegylated liposomal doxorubicin: In a study of 11 patients, 4 patients achieved an objective response and 7 patients had stable disease.[25] In a series of five patients, a median progression-free interval of 29 months was reported.[26]
- Hydroxyurea: A retrospective analysis reported the results of 16 children with previously treated desmoid tumors who were treated with hydroxyurea. Before hydroxyurea, seven patients had tumor progression, two patients had increased pain, and seven patients had both. Tumor shrinkage occurred in 37.5% of patients (with 18.7% partial remissions), and symptom improvement occurred in 68.7% of patients.[27]
- Vinorelbine: A retrospective review of 24 patients with desmoid-type fibromatosis (median age, 13.9 years; range, 1–23 years) received oral vinorelbine at eight centers of the Société Française des Cancers de l'Enfant between 2005 and 2020. For the 23 evaluable patients, 13% had partial responses, 78% had disease stabilization, and 9% had disease progression. The progression-free survival (PFS) rate was 89.3% at 24 months.[28]

##### Tyrosine kinase inhibitors

Targeted therapy has been used to treat children and adults with desmoid-type fibromatosis.

Evidence (sorafenib):

1. An international, prospective, phase III, double-blind study was conducted through the National Clinical Trials Network to evaluate the efficacy of sorafenib in patients with unresectable progressive or symptomatic desmoid tumors. Eighty-seven patients were enrolled (aged 18–72 years). Patients were randomly assigned in a 2:1 fashion to receive either sorafenib or placebo. Crossover to sorafenib was permitted after disease progression.[2][Level of evidence B1]
  - The objective response rate was 33% (95% confidence interval [CI], 20%–48%) in the sorafenib arm and 20% (95% CI, 8%–38%) in the placebo arm.
  - The median time to objective response was 9.5 months for patients treated with sorafenib and 13.3 months for patients who received the placebo.
  - The 2-year PFS rate was 81% for patients treated with sorafenib, compared with 36% for patients who received the placebo.

Evidence (pazopanib):

1. One small series included six patients (aged 3–21 years) with desmoid-type fibromatosis who were treated with pazopanib.[29]
  - Symptomatic improvement and stable disease were reported in all patients.
2. A randomized noncomparative study included adult patients with desmoid tumors who were treated with either pazopanib or methotrexate/vinblastine.[30]
  - About 84% of the patients who received pazopanib had no progression at 6 months.

##### NOTCH pathway/gamma-secretase inhibitors

The NOTCH pathway has been implicated in the development of desmoid tumors.[31] The NOTCH pathway/gamma-secretase inhibitor nirogacestat has been evaluated in adult and pediatric patients.

Evidence (nirogacestat):

1. One study included 17 adult patients with desmoid tumors, 15 of whom had variants in the APC or CTNNB1 genes.[32][Level of evidence C3]
  - Five patients (29%) achieved a confirmed partial response to nirogacestat.
  - Four adult patients experienced grade 1 irregular menstruation.
  - In a clinical trial (NCT03785964 (https://www.cancer.gov/clinicaltrials/NCT03785964)), 75% of women of childbearing potential reported events related to ovarian dysfunction.[33]
2. A small series included four patients younger than 20 years who received nirogacestat on a compassionate basis.[34][Level of evidence C3]
  - Three patients had a durable benefit, defined as a complete response (n = 1), partial response (n = 1), or stable disease (n = 1).
  - No patients experienced grades 3 or 4 adverse events.
3. The U.S. Food and Drug Administration (FDA) approved nirogacestat for the treatment of patients aged 18 years and older with progressive desmoid tumors who require systemic therapy. The approval was based on a prospective, randomized, placebo-controlled trial conducted by a consortium.[33]
  - In 142 patients, nirogacestat had a significant PFS benefit over placebo (hazard ratio for disease progression or death, 0.29; 95% CI, 0.15–0.55; P < .001).
  - The likelihood of being event free at 2 years was 76% with nirogacestat and 44% with placebo.
  - Nirogacestat was associated with significant benefits related to PFS, objective response, pain, symptom burden, physical functioning, role functioning, and health-related quality of life in adults with progressing desmoid tumors.
  - Nirogacestat was associated with a significant risk of ovarian failure.

##### NSAIDs

NSAIDs such as sulindac have been used in single cases for desmoid-type fibromatosis. The responses seen were usually disease stabilization.[35]

##### Antiestrogen treatment

Antiestrogen treatment, usually tamoxifen, plus sulindac has also resulted in disease stabilization.[36] A prospective trial of the combination of tamoxifen and sulindac reported few side effects, although asymptomatic ovarian cysts were common in girls. This combination showed relatively little activity, as measured by rates of response and PFS.[37][Level of evidence B4]

##### Surgery

Surgical resection should be used judiciously in patients with desmoid tumors because spontaneous regression can occur in up to 20% of cases. Surgical resection is recommended when tumor enlargement threatens the airway or when symptoms such as pain are persistent. A watch-and-wait strategy is otherwise preferred.

If surgery is chosen, the intent is to achieve clear margins. However, a retrospective review of children who underwent surgery for desmoid-type fibromatosis at St. Jude Children’s Research Hospital (SJCRH) reported no correlation between surgical margins and risk of recurrence.[19] In this study, 10 of 39 patients experienced a recurrence after surgery, with a median interval time of 2.5 years.

##### Radiation therapy

Radiation has been used for unresectable and symptomatic desmoid-type fibromatosis or postoperatively for tumors with inadequate resections if progression would have morbid consequences. The potential long-term complications of radiation therapy, especially subsequent neoplasms, make this modality less appealing in younger patients.[38]

Postoperative radiation therapy can be considered when recurrence or progression would entail additional surgery that might cause functional or cosmetic compromise and if radiation is considered acceptable in terms of morbidities.

#### Treatment options under clinical evaluation

Information about National Cancer Institute (NCI)-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

### Dermatofibrosarcoma Protuberans NOS

Dermatofibrosarcoma is a rare tumor that can be present in all age groups, but many of the reported cases arise in children.[39-41] A review of 451 cases in children younger than 20 years in the SEER Program database found that the incidence was 1 case per 1 million. The incidence was highest among Black patients aged 15 to 19 years. The most common sites were the trunk and extremities, which is similar to what is found in adults.

Ninety-five percent of patients underwent surgery. The overall survival (OS) rate was 100% at 5 years, 98% at 15 years, and 97% at 30 years. Male patients had decreased survival compared with female patients (P < .05).[42][Level of evidence C1]

#### Genomic alterations

The tumor has a consistent chromosomal translocation t(17;22)(q22;q13) that juxtaposes the COL1A1 gene with the PDGFRB gene.

#### Treatment of dermatofibrosarcoma protuberans

Guidelines for workup and management of dermatofibrosarcoma protuberans have been published.[43]

Treatment options for dermatofibrosarcoma protuberans include the following:

1. Surgery with or without radiation therapy.
2. Targeted therapy (imatinib).

##### Surgery with or without radiation therapy

Most patients with dermatofibrosarcoma tumors can be cured by complete surgical resection. Wide excision with negative margins or Mohs/modified-Mohs surgery will prevent most tumors from recurring.[44] Despite the locally aggressive behavior of the tumor, lymph node or visceral metastasis rarely occurs.

Evidence (surgery):

1. The EpSSG prospective NRSTS 2005 (NCT00334854) (https://www.cancer.gov/clinicaltrials/NCT00334854) trial identified 46 patients with dermatofibrosarcoma protuberans.[45] The median age at diagnosis was 6.9 years (range, 0.4–17.5 years). All patients had localized disease, 93% of patients had small tumors (<5 cm), and 76% of patients had Intergroup Rhabdomyosarcoma Study (IRS) group I tumors.
  - All patients underwent up-front surgery, and 32 patients required two procedures.
  - There were 11 patients with IRS group II tumors, 2 of whom went on to have a local recurrence.
  - After a median follow-up of 49 months (range, 4.2–130.9 months), all patients were alive at the time of this report.
  - The 5-year EFS rate was 92.6% (95% CI, 78.8%–97.6%), and the OS rate was 100%.

In retrospective reviews, postoperative radiation therapy after incomplete excision may have decreased the likelihood of recurrence.[46,47] Metastatic disease is more likely after multiple recurrences, and radiation or other adjuvant therapy should be considered in patients with recurrences that cannot be managed surgically.[40,42]

##### Targeted therapy (imatinib)

When surgical resection cannot be accomplished or the tumor is recurrent, treatment with imatinib (a tyrosine kinase inhibitor) has been effective in adult patients.[48-50]

Evidence (imatinib):

1. A systematic review of nine studies examined 152 adult patients with histologically proven dermatofibrosarcoma protuberans who were treated with imatinib.[51]
  - The study demonstrated a complete response rate of 5.2%, a partial response rate of 55.2%, and a stable disease rate of 27.6%.
  - There were no differences in the response rates based on imatinib dosing of either 400 mg or 800 mg per day.

### Inflammatory Myofibroblastic Tumor and Epithelioid Inflammatory Myofibroblastic Sarcoma

Inflammatory myofibroblastic tumor is a rare mesenchymal tumor that is more common in children and adolescents.[52-54]

#### Clinical presentation

Inflammatory myofibroblastic tumors are rare tumors that affect soft tissues and visceral organs of children and young adults.[55] They rarely metastasize but tend to be locally invasive. Usual anatomical sites of disease include soft tissue, lungs, spleen, colon, and breast.[52] A review of 42 cases of pediatric inflammatory myofibroblastic tumor of the bladder was published in 2015.[56]

Epithelioid inflammatory myofibroblastic sarcoma is an uncommon subtype of inflammatory myofibroblastic tumors that shows a male predominance and can present from infancy through adulthood.[57-59] This subtype shows epithelioid morphology and a perinuclear or nuclear membrane pattern of immunostaining for ALK.[57] The most common site of presentation is the abdomen, although other primary sites have been reported.[57-59]

#### Genomic alterations

Roughly one-half of inflammatory myofibroblastic tumors exhibit a clonal variant that activates the ALK gene (encodes a receptor tyrosine kinase) at chromosome 2p23.[60]

Most cases of epithelioid inflammatory myofibroblastic sarcoma have RANBP2::ALK gene fusions. RRBP1::ALK gene fusions have also been reported.[57-59] Because RANBP2 localizes to the nuclear pore, this likely explains the perinuclear or nuclear membrane pattern of staining noted for ALK in epithelioid inflammatory myofibroblastic sarcoma.

ROS1 and PDGFRB kinase fusions were identified in 8 of 11 patients (73%) who were negative for ALK by immunohistochemistry.[61][Level of evidence C3]

#### Prognosis

Inflammatory myofibroblastic tumors recur frequently but are rarely metastatic.[52-54] Studies of children with inflammatory myofibroblastic tumor show 5-year survival rates higher than 80%.[62]

Epithelioid inflammatory myofibroblastic sarcoma is an aggressive tumor that is generally treated with surgery. Before the availability of ALK inhibitors, disease progression and high mortality rates were common.[57,58,63] Epithelioid inflammatory myofibroblastic sarcoma generally responds to ALK inhibitors but progression on therapy has been observed, which is consistent with the aggressive clinical behavior of the tumor.[59]

#### Treatment of inflammatory myofibroblastic tumor

Treatment options for inflammatory myofibroblastic tumor include the following:

1. Surgery and chemotherapy.
2. Steroid therapy or NSAID therapy.
3. Targeted therapy (ALK inhibitors).

##### Surgery and chemotherapy

Complete surgical removal, when feasible, is the mainstay of therapy.[64]

Evidence (surgery with or without chemotherapy):

1. In a series of nine patients, the following was observed:[65][Level of evidence C1]
  - Four patients achieved continuous remission after complete resection.
  - Three patients with residual disease experienced disease recurrence but later achieved continuous remission.
  - One patient with metastatic disease responded to multiagent chemotherapy.
2. In another study of 31 patients who underwent complete surgical resection, 4 patients had local disease recurrences.[62]
  - Of the 4 patients with local recurrences, all patients were alive after surgical re-resection (3 patients) or adjuvant chemotherapy and resection (1 patient).
3. A review of German studies identified 37 patients younger than 21 years with inflammatory myofibroblastic tumors.[66][Level of evidence C1]
  - Of 20 patients, 17 had complete resections with no recurrences. Surgical resections can be limited to those procedures that preserve form and function.
  - All other patients were treated with a combination of surgery and various chemotherapy regimens.
  - The overall 5-year EFS rate was 75%, and the OS rate was 91%.
4. A series of 32 patients aged 18 years and younger found that complete excision was the mainstay of therapy, although some patients were treated with steroids or cytotoxic chemotherapy.[67][Level of evidence C1]
  - The OS rate was 94%.
  - Three patients had relapsed disease, two of whom died of the disease.
  - When complete excision was performed, with or without other treatments such as steroids, there was a high survival rate for these patients.

The benefit of chemotherapy has been noted in case reports.[68] A prospective registry of children with inflammatory myofibroblastic tumor from the EpSSG (2005–2016) found an EFS rate of 82.9% and an OS rate of 98.1% at 5 years in all patients. The response rate for patients who received systemic therapy (chemotherapy or ALK inhibitor therapy) was 63% when used as front-line therapy and 66% when used as second-line therapy. Eight of ten patients who received vinblastine and low-dose methotrexate and all five patients who received ALK inhibitors (all of whom had ALK-positive tumors) responded to treatment.[62]

A retrospective, international, multicenter study analyzed patients younger than 21 years with ROS1-altered inflammatory myofibroblastic tumors who were enrolled in either the EpSSG NRSTS-2005 study or the Soft Tissue Sarcoma Registry. Primary surgery was recommended if a microscopic radical resection without disfigurement was feasible. Of the 19 patients, 12 received neoadjuvant systemic therapy as first-line treatment (high-dose steroids, n = 2; vinorelbine/vinblastine with methotrexate, n = 6; ROS1 inhibitors, n = 8). With a median follow-up of 2.8 years, seven patients had an event. The 3-year EFS rate was 41% (95% CI, 11%–71%), and the OS rate was 100%. While many patients in this series received crizotinib, the specific ROS1 inhibitor used for each patient was not specified.[69]

##### Steroid therapy or NSAID therapy

There are case reports of response to either steroids or NSAIDs.[62,70,71]

##### Targeted therapy (ALK inhibitors)

Inflammatory myofibroblastic tumors respond to ALK inhibitor therapy, as follows:

Crizotinib

Evidence (crizotinib):

1. For pediatric patients with measurable disease, the use of crizotinib achieved partial tumor responses in three of six patients with ALK-translocated inflammatory myofibroblastic tumors.[72]
2. A case report of a patient aged 16 years with metastatic/multifocal ALK-positive inflammatory myofibroblastic tumor demonstrated a complete response and a 3-year disease-free interval with crizotinib therapy.[73]
3. One study included 14 patients with inflammatory myofibroblastic tumors who were treated with crizotinib.[74][Level of evidence C3]
  - Five patients had complete responses, seven had partial responses, and the remaining two had stable disease.
  - No patient had relapsed disease at the time the article was published.
4. Two adult patients with ALK-rearranged inflammatory myofibroblastic tumor achieved partial responses with crizotinib.[75][Level of evidence C3]
5. An extensive review confirmed the effectiveness of crizotinib in children with inflammatory myofibroblastic tumors in various locations.[76]

The FDA approved crizotinib for patients aged 1 year and older with unresectable, recurrent, or refractory inflammatory ALK-positive myofibroblastic tumors.

Ceritinib

Evidence (ceritinib):

1. Two pediatric patients enrolled in a clinical trial responded to treatment with ceritinib.[77]
  - One patient had a complete response that was durable for multiple years on continuing therapy.
  - The other patient had a partial response when the drug was discontinued for severe liver and renal toxicity.
2. In a multicenter phase I study of ceritinib, 7 of 10 patients with inflammatory myofibroblastic tumor had objective responses to ceritinib.[78]
3. In a phase I trial of ceritinib for adult patients who were previously treated with ALK inhibitors, one patient with inflammatory myofibroblastic tumor had a partial response.[79]

Alectinib

A case report described the successful treatment of a patient with an inflammatory myofibroblastic tumor and a FN1::ALK gene fusion using alectinib, a second-generation ALK inhibitor.[80]

For information about the treatment of this tumor in the lungs, see Childhood Pulmonary Inflammatory Myofibroblastic Tumors Treatment.

### Infantile Fibrosarcoma

There are two distinct types of fibrosarcoma in children and adolescents, as follows:

1. Infantile fibrosarcoma is a malignant fibroblastic tumor usually characterized by ETV6::NTRK3 gene fusions.
2. Adult-type fibrosarcoma is composed of monomorphic fibroblastic tumor cells. Some of the genomic features of adult-type fibrosarcoma have been recently described.[81]

These are two distinct pathological diagnoses and require different treatments.

#### Clinical presentation

Infantile fibrosarcoma usually occurs in children younger than 1 year. This tumor usually presents with a rapidly growing mass, often noted at birth or even seen in the prenatal ultrasound. The tumors are frequently quite large at the time of presentation.[82] Hypercalcemia secondary to elevated levels of parathyroid hormone–related protein has been reported as a presenting feature of this disease in newborns.[83]

These tumors have a low incidence of metastases at diagnosis.

#### Genomic alterations

The tumor usually has a characteristic cytogenetic translocation t(12;15)(p13;q25) to create the ETV6::NTRK3 fusion gene. Infantile fibrosarcoma shares this translocation and a virtually identical histological appearance with mesoblastic nephroma.

Infantile fibrosarcoma occasionally occurs in children up to age 4 years. A tumor with similar morphology has been identified in older children. In these older children, the tumors do not have the ETV6::NTRK3 fusion that is characteristic of the tumors in younger patients.[84] BRAF intragenic deletions have been described in cases of infantile fibrosarcoma. Some of these tumors also contained NTRK3 fusions.[85] One study described four young children (aged 2–10 years) with tumors that were histologically classified as infantile fibrosarcoma and had ALK rearrangements.[86]

The Associazione Italiana Ematologia Oncologia Pediatrica analyzed a cohort of 44 pediatric patients with tumors classified as infantile fibrosarcomas/congenital mesoblastic nephromas. Eight infantile fibrosarcoma–like mesenchymal tumors found to be negative for the ETV6::NTRK3 fusion gene were analyzed by RNA sequencing to identify novel driver events. They identified three fusion genes involving RAF1: GOLGA4::RAF1, LRRFIP2::RAF1, and CLIP1::RAF1. The three fusion proteins retained the entire catalytic domain of the RAF1 kinase.[87]

#### Treatment of infantile fibrosarcoma

Treatment options for infantile fibrosarcoma include the following:

1. Surgery, observation, and/or chemotherapy.
2. Targeted therapy.

##### Surgery, observation, and/or chemotherapy

Complete resection is curative in most patients with infantile fibrosarcoma. However, the large size of the lesion frequently makes resection without major functional consequences impossible. For instance, tumors of the extremities often require amputation for complete excision.

The European pediatric group has reported that observation may also be an option in patients with microscopic residual disease after surgery.[88] Twelve patients with microscopic residual disease received no further therapy and two patients experienced disease relapse. One patient obtained a complete remission after chemotherapy. Postoperative chemotherapy was administered to patients with higher group disease and those who progressed. In a subsequent study, only one of seven patients with microscopic residual disease progressed during observation. That patient achieved complete remission with chemotherapy.[89][Level of evidence C1]

Preoperative chemotherapy has made a more conservative surgical approach possible. Agents active in this setting include vincristine, dactinomycin, cyclophosphamide, and ifosfamide.[90,91]; [89,92,93][Level of evidence C1] Three older studies of patients with infantile fibrosarcoma suggested that an alkylator-free regimen was effective and used as the first treatment choice in patients with macroscopic disease.[88,89,94] However, newer results of studies using NTRK inhibitors have suggested that kinase inhibitors are an appropriate initial therapy.

##### Targeted therapy

Larotrectinib

Larotrectinib is an oral ATP-competitive inhibitor of TRK A, B, and C.

Evidence (larotrectinib):

1. A phase I/II trial of larotrectinib was completed in patients with recurrent infantile fibrosarcoma who harbored an NTRK gene fusion.[95]
  - Durable objective responses were seen in all eight patients, and responses occurred at a median of 1.7 months.
  - Most toxicities were grades 1 and 2, which included transaminitis, leukopenia, neutropenia, and vomiting. There were no grade 4 or grade 5 events attributed to larotrectinib.
2. In another study, three of five patients who achieved a partial response after neoadjuvant larotrectinib underwent a complete surgical resection with negative margins.[96,97]; [98][Level of evidence C2]
  - These three patients achieved an excellent pathological response (>98% treatment effect) and remained disease free 7 to 15 months after surgery.
3. In a follow-up report, 159 patients with TRK fusion–positive tumors were enrolled in three phase I/II trials. There were 28 patients with infantile fibrosarcoma who were treated with single-agent larotrectinib.[99][Level of evidence C2]
  - The response rate was 96%.
4. The Children’s Oncology Group conducted a phase II histology-agnostic trial of larotrectinib in children with NTRK fusion–positive solid tumors.[100] The study enrolled 33 patients, 18 with infantile fibrosarcoma and 15 with other solid tumors.
  - The overall response rate within six cycles was 94% (17 of 18; 95% adjusted CI, 72.7%–98.6%) for children with infantile fibrosarcoma and 60% (9 of 15; 95% CI, 32.3%–83.7%) for children with other solid tumors.
  - Six percent (2 of 33; 95% CI, 0.7%–22.2%) of patients developed progressive disease while on therapy.
  - The 2-year EFS and OS rates among these groups were 82.2% (95% CI, 54.3%–93.9%) and 93.8% (95% CI, 63.2%–99.1%) for infantile fibrosarcoma and 80% (95% CI, 50.0%–93.1%) and 93.3% (95% CI, 61.3%–99.0%) for other solid tumors, respectively.
  - Patients who underwent surgical resection of their tumor had prolonged EFS, with only 1 of these 16 patients experiencing disease progression.

Other TRK inhibitors

- LOXO-195: In a clinical trial, 1 of 8 pediatric patients with an ETV6::NTRK3–rearranged infantile fibrosarcoma developed progressive disease after 8 months of larotrectinib therapy and was found to have an acquired G623R resistance variant. The patient was treated with LOXO-195, a selective TRK inhibitor designed to overcome acquired resistance mediated by recurrent kinase domain variants. The patient experienced a transient partial response.[101] LOXO-195 is no longer being developed.

VEGFR inhibitor

- Pazopanib: A patient aged 2 months with infantile fibrosarcoma was initially treated with chemotherapy. At disease progression, a response was seen with pazopanib therapy.[102]

#### Treatment options under clinical evaluation

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

### Fibrosarcoma NOS

These tumors lack the translocation seen in infantile fibrosarcomas. They present like most nonrhabdomyosarcomas, and the management approach is similar.

### Myxofibrosarcoma

Myxofibrosarcoma is a rare lesion, especially in childhood. It is typically treated with complete surgical resection.

### Low-Grade Fibromyxoid Sarcoma

Low-grade fibromyxoid sarcoma is a histologically deceptive soft tissue neoplasm that most commonly affects young and middle-aged adults. It is commonly located deep within the extremities.[103-105]

A Children's Oncology Group (COG) trial (ARST0332 [NCT00346164] (https://www.cancer.gov/clinicaltrials/NCT00346164)) enrolled 11 patients with this tumor type. The median age at diagnosis was 13 years, and males were more commonly affected. The most common tumor sites were the lower and upper extremities (n = 9). None of the patients developed local or distant disease recurrence at a median follow up of 2.7 years.[106]

#### Genomic alterations

Low-grade fibromyxoid sarcoma is characterized by a FUS::CREB3L2 gene translocation and, rarely, alternative gene translocations such as FUS::CREB3L1 and EWSR1::CREB3L1.[107,108]

#### Prognosis

In a review of 33 patients (3 were younger than 18 years) with low-grade fibromyxoid sarcoma, 21 patients developed a local recurrence after intervals of up to 15 years (median, 3.5 years). Fifteen patients developed metastases up to 45 years (median, 5 years) from diagnosis, most commonly to the lungs and pleura. This finding emphasizes the need for continued follow-up of these patients.[103] Even after metastases occur, the disease course may be indolent.[109]

In another report, 14 of 73 patients were younger than 18 years. In this series with a relatively short follow-up (median of 24 months), only 8 of 54 patients with adequate follow-up developed local (9%) or distant (6%) disease recurrence. This report suggested that the behavior of this tumor might be significantly better than previously reported.[110] However, because late metastases can occur, careful monitoring of these patients is warranted.

A study by the Ultra-Rare Sarcoma Working Group examined 32 patients with rare occurrences of distant metastases (20 with metastases at diagnosis, 12 after initial resection). Most metastases occurred in the lungs. Treatments varied, and minimal responses were observed to anthracycline-based and gemcitabine-based regimens with trabectidin. However, there were few patients in each treatment group.[111]

#### Treatment of low-grade fibromyxoid sarcoma

Treatment options for low-grade fibromyxoid sarcoma include the following:

1. Surgery.

Low-grade fibromyxoid sarcoma is not very chemosensitive, and the limited treatment information suggests that surgery is the treatment of choice.[109]

Evidence (surgery):

1. The German Cooperative Weichteilsarkom Studiengruppe (CWS) reported study results for 31 patients younger than 21 years with low-grade fibromyxoid sarcoma.[104][Level of evidence C2]
  - The 5-year EFS rate was 71% (95% CI, ±18.6%), the 5-year local relapse-free survival rate was 76% (95% CI, ±17.6%), and the 5-year OS rate was 100%.
  - Among 24 patients who had R0 resections (complete resection with negative microscopic margins), 5 patients (21%) experienced disease relapses (3 local, 1 metastatic, and 1 combined).
  - Among seven patients who had R1 resections (margins were microscopically positive), three patients (43%) experienced local disease relapses.

There are little data regarding the use of chemotherapy and/or radiation therapy in this disease. One report suggests that trabectedin may be effective in the treatment of low-grade fibromyxoid sarcoma.[112]

### Sclerosing Epithelioid Fibrosarcoma

Sclerosing epithelioid fibrosarcoma is a rare malignant sarcoma that commonly harbors EWSR1 gene fusions and has an aggressive clinical course. The tumor responds poorly to chemotherapy.[113,114]

#### Genomic characteristics

Sclerosing epithelioid fibrosarcoma most commonly has the EWSR1::CREB3L1 gene fusion. However, EWSR1 may have other partners, including CREB3L2 and CREB3L3.[115,116] Gene fusions involving FUS (including the FUS::CREB3L2 fusion associated with low-grade fibromyxoid sarcoma) and PAX5 (e.g., PAX5::CREB3L1) are uncommon but can occur.[116,117] For cases of sclerosing epithelioid fibrosarcoma that lack MUC4 expression, EWSR1 gene fusions are generally absent, while a gene fusion involving YAP1 and KMT2A is commonly observed.[113,115,118,119] Sclerosing epithelioid fibrosarcoma has more structural and chromosomal segmental alterations than low-grade fibromyxoid fibrosarcoma.[115]

#### Treatment of sclerosing epithelioid fibrosarcoma

Treatment options for sclerosing epithelioid fibrosarcoma include the following:

1. Surgery.

The tumor responds poorly to chemotherapy.[120] Therefore, it is typically treated with complete surgical excision. Long-term follow-up is recommended because late local recurrences and metastases can occur.

### References

Lewis JJ, Boland PJ, Leung DH, et al.: The enigma of desmoid tumors. Ann Surg 229 (6): 866-72; discussion 872-3, 1999.10363901
Gounder MM, Mahoney MR, Van Tine BA, et al.: Sorafenib for Advanced and Refractory Desmoid Tumors. N Engl J Med 379 (25): 2417-2428, 2018.30575484
Nieuwenhuis MH, Casparie M, Mathus-Vliegen LM, et al.: A nation-wide study comparing sporadic and familial adenomatous polyposis-related desmoid-type fibromatoses. Int J Cancer 129 (1): 256-61, 2011.20830713
Lazar AJ, Tuvin D, Hajibashi S, et al.: Specific mutations in the beta-catenin gene (CTNNB1) correlate with local recurrence in sporadic desmoid tumors. Am J Pathol 173 (5): 1518-27, 2008.18832571
Rossato M, Rigotti M, Grazia M, et al.: Congenital hypertrophy of the retinal pigment epithelium (CHRPE) and familial adenomatous polyposis (FAP). Acta Ophthalmol Scand 74 (4): 338-42, 1996.8883546
Baker RH, Heinemann MH, Miller HH, et al.: Hyperpigmented lesions of the retinal pigment epithelium in familial adenomatous polyposis. Am J Med Genet 31 (2): 427-35, 1988.2852900
Kattentidt Mouravieva AA, Geurts-Giele IR, de Krijger RR, et al.: Identification of Familial Adenomatous Polyposis carriers among children with desmoid tumours. Eur J Cancer 48 (12): 1867-74, 2012.22305464
Wang WL, Nero C, Pappo A, et al.: CTNNB1 genotyping and APC screening in pediatric desmoid tumors: a proposed algorithm. Pediatr Dev Pathol 15 (5): 361-7, 2012 Sep-Oct.22372443
Baday YI, Navai SA, Hicks MJ, et al.: Pediatric liposarcoma: A case series and literature review. Pediatr Blood Cancer 68 (12): e29327, 2021.34520106
Merchant NB, Lewis JJ, Woodruff JM, et al.: Extremity and trunk desmoid tumors: a multifactorial analysis of outcome. Cancer 86 (10): 2045-52, 1999.10570430
Faulkner LB, Hajdu SI, Kher U, et al.: Pediatric desmoid tumor: retrospective analysis of 63 cases. J Clin Oncol 13 (11): 2813-8, 1995.7595743 96067242
Honeyman JN, Theilen TM, Knowles MA, et al.: Desmoid fibromatosis in children and adolescents: a conservative approach to management. J Pediatr Surg 48 (1): 62-6, 2013.23331794
Bonvalot S, Ternès N, Fiore M, et al.: Spontaneous regression of primary abdominal wall desmoid tumors: more common than previously thought. Ann Surg Oncol 20 (13): 4096-102, 2013.24052312
Bonvalot S, Eldweny H, Haddad V, et al.: Extra-abdominal primary fibromatosis: Aggressive management could be avoided in a subgroup of patients. Eur J Surg Oncol 34 (4): 462-8, 2008.17709227
Merchant TE, Nguyen D, Walter AW, et al.: Long-term results with radiation therapy for pediatric desmoid tumors. Int J Radiat Oncol Biol Phys 47 (5): 1267-71, 2000.10889380 20349474
Zelefsky MJ, Harrison LB, Shiu MH, et al.: Combined surgical resection and iridium 192 implantation for locally advanced and recurrent desmoid tumors. Cancer 67 (2): 380-4, 1991.1985733 91091771
Weiss AJ, Lackman RD: Low-dose chemotherapy of desmoid tumors. Cancer 64 (6): 1192-4, 1989.2766217 89354167
Klein WA, Miller HH, Anderson M, et al.: The use of indomethacin, sulindac, and tamoxifen for the treatment of desmoid tumors associated with familial polyposis. Cancer 60 (12): 2863-8, 1987.2824015 88052481
Soto-Miranda MA, Sandoval JA, Rao B, et al.: Surgical treatment of pediatric desmoid tumors. A 12-year, single-center experience. Ann Surg Oncol 20 (11): 3384-90, 2013.23838914
Desmoid Tumor Working Group: The management of desmoid tumours: A joint global consensus-based guideline approach for adult and paediatric patients. Eur J Cancer 127: 96-107, 2020.32004793
Penel N, Le Cesne A, Bonvalot S, et al.: Surgical versus non-surgical approach in primary desmoid-type fibromatosis patients: A nationwide prospective cohort from the French Sarcoma Group. Eur J Cancer 83: 125-131, 2017.28735069
Orbach D, Brennan B, Bisogno G, et al.: The EpSSG NRSTS 2005 treatment protocol for desmoid-type fibromatosis in children: an international prospective case series. Lancet Child Adolesc Health 1 (4): 284-292, 2017.30169184
Skapek SX, Ferguson WS, Granowetter L, et al.: Vinblastine and methotrexate for desmoid fibromatosis in children: results of a Pediatric Oncology Group Phase II Trial. J Clin Oncol 25 (5): 501-6, 2007.17290057
Gega M, Yanagi H, Yoshikawa R, et al.: Successful chemotherapeutic modality of doxorubicin plus dacarbazine for the treatment of desmoid tumors in association with familial adenomatous polyposis. J Clin Oncol 24 (1): 102-5, 2006.16382119
Constantinidou A, Jones RL, Scurr M, et al.: Pegylated liposomal doxorubicin, an effective, well-tolerated treatment for refractory aggressive fibromatosis. Eur J Cancer 45 (17): 2930-4, 2009.19767198
Ananth P, Werger A, Voss S, et al.: Liposomal doxorubicin: Effective treatment for pediatric desmoid fibromatosis. Pediatr Blood Cancer 64 (7): , 2017.27905688
Ferrari A, Orbach D, Affinita MC, et al.: Evidence of hydroxyurea activity in children with pretreated desmoid-type fibromatosis: A new option in the armamentarium of systemic therapies. Pediatr Blood Cancer 66 (1): e27472, 2019.30270493
Kornreich L, Orbach D, Nicolas N, et al.: Oral vinorelbine in young patients with desmoid-type fibromatosis. Tumori 109 (5): 511-518, 2023.37114926
Agresta L, Kim H, Turpin BK, et al.: Pazopanib therapy for desmoid tumors in adolescent and young adult patients. Pediatr Blood Cancer 65 (6): e26968, 2018.29384266
Toulmonde M, Pulido M, Ray-Coquard I, et al.: Pazopanib or methotrexate-vinblastine combination chemotherapy in adult patients with progressive desmoid tumours (DESMOPAZ): a non-comparative, randomised, open-label, multicentre, phase 2 study. Lancet Oncol 20 (9): 1263-1272, 2019.31331699
Shang H, Braggio D, Lee YJ, et al.: Targeting the Notch pathway: A potential therapeutic approach for desmoid tumors. Cancer 121 (22): 4088-96, 2015.26349011
Kummar S, O'Sullivan Coyne G, Do KT, et al.: Clinical Activity of the γ-Secretase Inhibitor PF-03084014 in Adults With Desmoid Tumors (Aggressive Fibromatosis). J Clin Oncol 35 (14): 1561-1569, 2017.28350521
Gounder M, Ratan R, Alcindor T, et al.: Nirogacestat, a γ-Secretase Inhibitor for Desmoid Tumors. N Engl J Med 388 (10): 898-912, 2023.36884323
Takahashi T, Prensner JR, Robson CD, et al.: Safety and efficacy of gamma-secretase inhibitor nirogacestat (PF-03084014) in desmoid tumor: Report of four pediatric/young adult cases. Pediatr Blood Cancer 67 (10): e28636, 2020.32762028
Meazza C, Bisogno G, Gronchi A, et al.: Aggressive fibromatosis in children and adolescents: the Italian experience. Cancer 116 (1): 233-40, 2010.19950127
Hansmann A, Adolph C, Vogel T, et al.: High-dose tamoxifen and sulindac as first-line treatment for desmoid tumors. Cancer 100 (3): 612-20, 2004.14745880
Skapek SX, Anderson JR, Hill DA, et al.: Safety and efficacy of high-dose tamoxifen and sulindac for desmoid tumor in children: results of a Children's Oncology Group (COG) phase II study. Pediatr Blood Cancer 60 (7): 1108-12, 2013.23281268
Rutenberg MS, Indelicato DJ, Knapik JA, et al.: External-beam radiotherapy for pediatric and young adult desmoid tumors. Pediatr Blood Cancer 57 (3): 435-42, 2011.21744472
Buckley PG, Mantripragada KK, Benetkiewicz M, et al.: A full-coverage, high-resolution human chromosome 22 genomic microarray for clinical and research applications. Hum Mol Genet 11 (25): 3221-9, 2002.12444106
Valdivielso-Ramos M, Torrelo A, Campos M, et al.: Pediatric dermatofibrosarcoma protuberans in Madrid, Spain: multi-institutional outcomes. Pediatr Dermatol 31 (6): 676-82, 2014 Nov-Dec.25424208
Gooskens SL, Oranje AP, van Adrichem LN, et al.: Imatinib mesylate for children with dermatofibrosarcoma protuberans (DFSP). Pediatr Blood Cancer 55 (2): 369-73, 2010.20582941
Rubio GA, Alvarado A, Gerth DJ, et al.: Incidence and Outcomes of Dermatofibrosarcoma Protuberans in the US Pediatric Population. J Craniofac Surg 28 (1): 182-184, 2017.27922973
Miller SJ, Alam M, Andersen JS, et al.: Dermatofibrosarcoma protuberans. J Natl Compr Canc Netw 10 (3): 312-8, 2012.22393193
Meguerditchian AN, Wang J, Lema B, et al.: Wide excision or Mohs micrographic surgery for the treatment of primary dermatofibrosarcoma protuberans. Am J Clin Oncol 33 (3): 300-3, 2010.19858696
Brennan B, Zanetti I, De Salvo GL, et al.: Dermatofibrosarcoma protuberans in children and adolescents: The European Paediatric Soft Tissue Sarcoma Study Group prospective trial (EpSSG NRSTS 2005). Pediatr Blood Cancer 67 (10): e28351, 2020.32558231
Dagan R, Morris CG, Zlotecki RA, et al.: Radiotherapy in the treatment of dermatofibrosarcoma protuberans. Am J Clin Oncol 28 (6): 537-9, 2005.16317260
Sun LM, Wang CJ, Huang CC, et al.: Dermatofibrosarcoma protuberans: treatment results of 35 cases. Radiother Oncol 57 (2): 175-81, 2000.11054521
Price VE, Fletcher JA, Zielenska M, et al.: Imatinib mesylate: an attractive alternative in young children with large, surgically challenging dermatofibrosarcoma protuberans. Pediatr Blood Cancer 44 (5): 511-5, 2005.15503291
McArthur GA, Demetri GD, van Oosterom A, et al.: Molecular and clinical analysis of locally advanced dermatofibrosarcoma protuberans treated with imatinib: Imatinib Target Exploration Consortium Study B2225. J Clin Oncol 23 (4): 866-73, 2005.15681532
Rutkowski P, Van Glabbeke M, Rankin CJ, et al.: Imatinib mesylate in advanced dermatofibrosarcoma protuberans: pooled analysis of two phase II clinical trials. J Clin Oncol 28 (10): 1772-9, 2010.20194851
Navarrete-Dechent C, Mori S, Barker CA, et al.: Imatinib Treatment for Locally Advanced or Metastatic Dermatofibrosarcoma Protuberans: A Systematic Review. JAMA Dermatol 155 (3): 361-369, 2019.30601909
Kovach SJ, Fischer AC, Katzman PJ, et al.: Inflammatory myofibroblastic tumors. J Surg Oncol 94 (5): 385-91, 2006.16967468
Brodlie M, Barwick SC, Wood KM, et al.: Inflammatory myofibroblastic tumours of the respiratory tract: paediatric case series with varying clinical presentations. J Laryngol Otol 125 (8): 865-8, 2011.21481297
Xiao Y, Zhou S, Ma C, et al.: Radiological and histopathological features of hepatic inflammatory myofibroblastic tumour: analysis of 10 cases. Clin Radiol 68 (11): 1114-20, 2013.23876410
Karnak I, Senocak ME, Ciftci AO, et al.: Inflammatory myofibroblastic tumor in children: diagnosis and treatment. J Pediatr Surg 36 (6): 908-12, 2001.11381424
Collin M, Charles A, Barker A, et al.: Inflammatory myofibroblastic tumour of the bladder in children: a review. J Pediatr Urol 11 (5): 239-45, 2015.25982020
Mariño-Enríquez A, Wang WL, Roy A, et al.: Epithelioid inflammatory myofibroblastic sarcoma: An aggressive intra-abdominal variant of inflammatory myofibroblastic tumor with nuclear membrane or perinuclear ALK. Am J Surg Pathol 35 (1): 135-44, 2011.21164297
Lee JC, Li CF, Huang HY, et al.: ALK oncoproteins in atypical inflammatory myofibroblastic tumours: novel RRBP1-ALK fusions in epithelioid inflammatory myofibroblastic sarcoma. J Pathol 241 (3): 316-323, 2017.27874193
Trahair T, Gifford AJ, Fordham A, et al.: Crizotinib and Surgery for Long-Term Disease Control in Children and Adolescents With ALK-Positive Inflammatory Myofibroblastic Tumors. JCO Precis Oncol 3: , 2019.32914017
Coffin CM, Hornick JL, Fletcher CD: Inflammatory myofibroblastic tumor: comparison of clinicopathologic, histologic, and immunohistochemical features including ALK expression in atypical and aggressive cases. Am J Surg Pathol 31 (4): 509-20, 2007.17414097
Lovly CM, Gupta A, Lipson D, et al.: Inflammatory myofibroblastic tumors harbor multiple potentially actionable kinase fusions. Cancer Discov 4 (8): 889-95, 2014.24875859
Casanova M, Brennan B, Alaggio R, et al.: Inflammatory myofibroblastic tumor: The experience of the European pediatric Soft Tissue Sarcoma Study Group (EpSSG). Eur J Cancer 127: 123-129, 2020.32007712
Yu L, Liu J, Lao IW, et al.: Epithelioid inflammatory myofibroblastic sarcoma: a clinicopathological, immunohistochemical and molecular cytogenetic analysis of five additional cases and review of the literature. Diagn Pathol 11 (1): 67, 2016.27460384
Devaney KO, Lafeir DJ, Triantafyllou A, et al.: Inflammatory myofibroblastic tumors of the head and neck: evaluation of clinicopathologic and prognostic features. Eur Arch Otorhinolaryngol 269 (12): 2461-5, 2012.22588194
Mehta B, Mascarenhas L, Zhou S, et al.: Inflammatory myofibroblastic tumors in childhood. Pediatr Hematol Oncol 30 (7): 640-5, 2013.23988029
Kube S, Vokuhl C, Dantonello T, et al.: Inflammatory myofibroblastic tumors-A retrospective analysis of the Cooperative Weichteilsarkom Studiengruppe. Pediatr Blood Cancer 65 (6): e27012, 2018.29480552
Dalton BG, Thomas PG, Sharp NE, et al.: Inflammatory myofibroblastic tumors in children. J Pediatr Surg 51 (4): 541-4, 2016.26732283
Favini F, Resti AG, Collini P, et al.: Inflammatory myofibroblastic tumor of the conjunctiva: response to chemotherapy with low-dose methotrexate and vinorelbine. Pediatr Blood Cancer 54 (3): 483-5, 2010.19890966
Schoot RA, Orbach D, Minard Colin V, et al.: Inflammatory Myofibroblastic Tumor With ROS1 Gene Fusions in Children and Young Adolescents. JCO Precis Oncol 7: e2300323, 2023.37856763
Doski JJ, Priebe CJ, Driessnack M, et al.: Corticosteroids in the management of unresected plasma cell granuloma (inflammatory pseudotumor) of the lung. J Pediatr Surg 26 (9): 1064-6, 1991.1941485
Diop B, Konate I, Ka S, et al.: Mesenteric myofibroblastic tumor: NSAID therapy after incomplete resection. J Visc Surg 148 (4): e311-4, 2011.21872549
Mossé YP, Lim MS, Voss SD, et al.: Safety and activity of crizotinib for paediatric patients with refractory solid tumours or anaplastic large-cell lymphoma: a Children's Oncology Group phase 1 consortium study. Lancet Oncol 14 (6): 472-80, 2013.23598171
Gaudichon J, Jeanne-Pasquier C, Deparis M, et al.: Complete and Repeated Response of a Metastatic ALK-rearranged Inflammatory Myofibroblastic Tumor to Crizotinib in a Teenage Girl. J Pediatr Hematol Oncol 38 (4): 308-11, 2016.26808369
Mossé YP, Voss SD, Lim MS, et al.: Targeting ALK With Crizotinib in Pediatric Anaplastic Large Cell Lymphoma and Inflammatory Myofibroblastic Tumor: A Children's Oncology Group Study. J Clin Oncol 35 (28): 3215-3221, 2017.28787259
Butrynski JE, D'Adamo DR, Hornick JL, et al.: Crizotinib in ALK-rearranged inflammatory myofibroblastic tumor. N Engl J Med 363 (18): 1727-33, 2010.20979472
Nakano K: Inflammatory myofibroblastic tumors: recent progress and future of targeted therapy. Jpn J Clin Oncol 53 (10): 885-892, 2023.37394916
Brivio E, Zwaan CM: ALK inhibition in two emblematic cases of pediatric inflammatory myofibroblastic tumor: Efficacy and side effects. Pediatr Blood Cancer 66 (5): e27645, 2019.30697903
Fischer M, Moreno L, Ziegler DS, et al.: Ceritinib in paediatric patients with anaplastic lymphoma kinase-positive malignancies: an open-label, multicentre, phase 1, dose-escalation and dose-expansion study. Lancet Oncol 22 (12): 1764-1776, 2021.34780709
Nishio M, Murakami H, Horiike A, et al.: Phase I Study of Ceritinib (LDK378) in Japanese Patients with Advanced, Anaplastic Lymphoma Kinase-Rearranged Non-Small-Cell Lung Cancer or Other Tumors. J Thorac Oncol 10 (7): 1058-66, 2015.26020125
Fujiki T, Sakai Y, Ikawa Y, et al.: Pediatric inflammatory myofibroblastic tumor of the bladder with ALK-FN1 fusion successfully treated by alectinib. Pediatr Blood Cancer 70 (4): e30172, 2023.36635892
Gounder MM, Agaram NP, Trabucco SE, et al.: Clinical genomic profiling in the management of patients with soft tissue and bone sarcoma. Nat Commun 13 (1): 3406, 2022.35705558
Sulkowski JP, Raval MV, Browne M: Margin status and multimodal therapy in infantile fibrosarcoma. Pediatr Surg Int 29 (8): 771-6, 2013.23765394
Hirschfeld R, Welch JJG, Harrison DJ, et al.: Two cases of humoral hypercalcemia of malignancy complicating infantile fibrosarcoma. Pediatr Blood Cancer 64 (10): , 2017.28371408
Kao YC, Fletcher CDM, Alaggio R, et al.: Recurrent BRAF Gene Fusions in a Subset of Pediatric Spindle Cell Sarcomas: Expanding the Genetic Spectrum of Tumors With Overlapping Features With Infantile Fibrosarcoma. Am J Surg Pathol 42 (1): 28-38, 2018.28877062
Wegert J, Vokuhl C, Collord G, et al.: Recurrent intragenic rearrangements of EGFR and BRAF in soft tissue tumors of infants. Nat Commun 9 (1): 2378, 2018.29915264
Tan SY, Al-Ibraheemi A, Ahrens WA, et al.: ALK rearrangements in infantile fibrosarcoma-like spindle cell tumours of soft tissue and kidney. Histopathology 80 (4): 698-707, 2022.34843129
Motta M, Barresi S, Pizzi S, et al.: RAF1 gene fusions are recurrent driver events in infantile fibrosarcoma-like mesenchymal tumors. J Pathol 263 (2): 166-177, 2024.38629245
Orbach D, Rey A, Cecchetto G, et al.: Infantile fibrosarcoma: management based on the European experience. J Clin Oncol 28 (2): 318-23, 2010.19917847
Orbach D, Brennan B, De Paoli A, et al.: Conservative strategy in infantile fibrosarcoma is possible: The European paediatric Soft tissue sarcoma Study Group experience. Eur J Cancer 57: 1-9, 2016.26849118
Hawkins DS, Black JO, Orbach D, et al.: Nonrhabdomyosarcoma soft-tissue sarcomas. In: Blaney SM, Helman LJ, Adamson PC, eds.: Pizzo and Poplack's Pediatric Oncology. 8th ed. Wolters Kluwer, 2020, pp 721-46.
Loh ML, Ahn P, Perez-Atayde AR, et al.: Treatment of infantile fibrosarcoma with chemotherapy and surgery: results from the Dana-Farber Cancer Institute and Children's Hospital, Boston. J Pediatr Hematol Oncol 24 (9): 722-6, 2002.12468912 22356399
Akyüz C, Küpeli S, Varan A, et al.: Infantile fibrosarcoma: retrospective analysis of eleven patients. Tumori 97 (2): 166-9, 2011 Mar-Apr.21617710
Gallego S, Pericas N, Barber I, et al.: Infantile fibrosarcoma of the retroperitoneum: a site of unfavorable prognosis? Pediatr Hematol Oncol 28 (5): 451-3, 2011.21345076
Parida L, Fernandez-Pineda I, Uffman JK, et al.: Clinical management of infantile fibrosarcoma: a retrospective single-institution review. Pediatr Surg Int 29 (7): 703-8, 2013.23708972
Laetsch TW, DuBois SG, Mascarenhas L, et al.: Larotrectinib for paediatric solid tumours harbouring NTRK gene fusions: phase 1 results from a multicentre, open-label, phase 1/2 study. Lancet Oncol 19 (5): 705-714, 2018.29606586
Kummar S, Lassen UN: TRK Inhibition: A New Tumor-Agnostic Treatment Strategy. Target Oncol 13 (5): 545-556, 2018.30276762
Drilon A, Laetsch TW, Kummar S, et al.: Efficacy of Larotrectinib in TRK Fusion-Positive Cancers in Adults and Children. N Engl J Med 378 (8): 731-739, 2018.29466156
DuBois SG, Laetsch TW, Federman N, et al.: The use of neoadjuvant larotrectinib in the management of children with locally advanced TRK fusion sarcomas. Cancer 124 (21): 4241-4247, 2018.30204247
Hong DS, DuBois SG, Kummar S, et al.: Larotrectinib in patients with TRK fusion-positive solid tumours: a pooled analysis of three phase 1/2 clinical trials. Lancet Oncol 21 (4): 531-540, 2020.32105622
Laetsch TW, Voss S, Ludwig K, et al.: Larotrectinib for Newly Diagnosed Infantile Fibrosarcoma and Other Pediatric NTRK Fusion-Positive Solid Tumors (Children's Oncology Group ADVL1823). J Clin Oncol 43 (10): 1188-1197, 2025.39652801
Drilon A, Nagasubramanian R, Blake JF, et al.: A Next-Generation TRK Kinase Inhibitor Overcomes Acquired Resistance to Prior TRK Kinase Inhibition in Patients with TRK Fusion-Positive Solid Tumors. Cancer Discov 7 (9): 963-972, 2017.28578312
Yanagisawa R, Noguchi M, Fujita K, et al.: Preoperative Treatment With Pazopanib in a Case of Chemotherapy-Resistant Infantile Fibrosarcoma. Pediatr Blood Cancer 63 (2): 348-51, 2016.26375879
Evans HL: Low-grade fibromyxoid sarcoma: a clinicopathologic study of 33 cases with long-term follow-up. Am J Surg Pathol 35 (10): 1450-62, 2011.21921785
Scheer M, Vokuhl C, Veit-Friedrich I, et al.: Low-grade fibromyxoid sarcoma: A report of the Cooperative Weichteilsarkom Studiengruppe (CWS). Pediatr Blood Cancer 67 (2): e28009, 2020.31736251
Fletcher CDM, Bridge JA, Hogendoorn P, et al., eds.: WHO Classification of Tumours of Soft Tissue and Bone. 4th ed. IARC Press, 2013.
Sargar K, Kao SC, Spunt SL, et al.: MRI and CT of Low-Grade Fibromyxoid Sarcoma in Children: A Report From Children's Oncology Group Study ARST0332. AJR Am J Roentgenol 205 (2): 414-20, 2015.26204295
Guillou L, Benhattar J, Gengler C, et al.: Translocation-positive low-grade fibromyxoid sarcoma: clinicopathologic and molecular analysis of a series expanding the morphologic spectrum and suggesting potential relationship to sclerosing epithelioid fibrosarcoma: a study from the French Sarcoma Group. Am J Surg Pathol 31 (9): 1387-402, 2007.17721195
Mohamed M, Fisher C, Thway K: Low-grade fibromyxoid sarcoma: Clinical, morphologic and genetic features. Ann Diagn Pathol 28: 60-67, 2017.28648941
O'Sullivan MJ, Sirgi KE, Dehner LP: Low-grade fibrosarcoma (hyalinizing spindle cell tumor with giant rosettes) with pulmonary metastases at presentation: case report and review of the literature. Int J Surg Pathol 10 (3): 211-6, 2002.12232578
Folpe AL, Lane KL, Paull G, et al.: Low-grade fibromyxoid sarcoma and hyalinizing spindle cell tumor with giant rosettes: a clinicopathologic study of 73 cases supporting their identity and assessing the impact of high-grade areas. Am J Surg Pathol 24 (10): 1353-60, 2000.11023096
Giani C, Denu RA, Ljevar S, et al.: Low-grade fibromyxoid sarcoma and sclerosing epithelioid fibrosarcoma, outcome of advanced disease: retrospective study from the Ultra-Rare Sarcoma Working Group. ESMO Open 9 (9): 103689, 2024.39265219
Maretty-Nielsen K, Baerentzen S, Keller J, et al.: Low-Grade Fibromyxoid Sarcoma: Incidence, Treatment Strategy of Metastases, and Clinical Significance of the FUS Gene. Sarcoma 2013: 256280, 2013.23818812
Prieto-Granada C, Zhang L, Chen HW, et al.: A genetic dichotomy between pure sclerosing epithelioid fibrosarcoma (SEF) and hybrid SEF/low-grade fibromyxoid sarcoma: a pathologic and molecular study of 18 cases. Genes Chromosomes Cancer 54 (1): 28-38, 2015.25231134
Arbajian E, Puls F, Antonescu CR, et al.: In-depth Genetic Analysis of Sclerosing Epithelioid Fibrosarcoma Reveals Recurrent Genomic Alterations and Potential Treatment Targets. Clin Cancer Res 23 (23): 7426-7434, 2017.28939748
Arbajian E, Puls F, Magnusson L, et al.: Recurrent EWSR1-CREB3L1 gene fusions in sclerosing epithelioid fibrosarcoma. Am J Surg Pathol 38 (6): 801-8, 2014.24441665
Dewaele B, Libbrecht L, Levy G, et al.: A novel EWS-CREB3L3 gene fusion in a mesenteric sclerosing epithelioid fibrosarcoma. Genes Chromosomes Cancer 56 (9): 695-699, 2017.28569045
Porteus C, Gan Q, Gong Y, et al.: Sclerosing epithelioid fibrosarcoma: cytologic characterization with histologic, immunohistologic, molecular, and clinical correlation of 8 cases. J Am Soc Cytopathol 9 (6): 513-519, 2020 Nov - Dec.32624384
Puls F, Agaimy A, Flucke U, et al.: Recurrent Fusions Between YAP1 and KMT2A in Morphologically Distinct Neoplasms Within the Spectrum of Low-grade Fibromyxoid Sarcoma and Sclerosing Epithelioid Fibrosarcoma. Am J Surg Pathol 44 (5): 594-606, 2020.31913156
Warmke LM, Meis JM: Sclerosing Epithelioid Fibrosarcoma: A Distinct Sarcoma With Aggressive Features. Am J Surg Pathol 45 (3): 317-328, 2021.32769431
Chew W, Benson C, Thway K, et al.: Clinical Characteristics and efficacy of chemotherapy in sclerosing epithelioid fibrosarcoma. Med Oncol 35 (11): 138, 2018.30187231

## Treatment of Skeletal Muscle Tumors

Skeletal muscle tumors have several subtypes, including the following:

- Rhabdomyosarcoma.
- Ectomesenchymoma.

### Rhabdomyosarcoma

For more information, see Childhood Rhabdomyosarcoma Treatment.

### Ectomesenchymoma

Ectomesenchymoma is a rare skeletal muscle tumor that mainly occurs in children. It is a biphenotypic soft tissue sarcoma with both mesenchymal and ectodermal components.

A single-institution retrospective review identified seven cases of malignant ectomesenchymoma.[1] All seven patients were male, with a mean age of 7.5 months (range, 0.6–17.0 months). Five of the seven patients in this series were healthy and free of disease at the time of reporting.

#### Histological features and genomic alterations

A retrospective review of six patients with malignant ectomesenchymoma from a single institution identified rhabdomyosarcoma as the mesenchymal element in five of six tumors.[2] Tumors with an alveolar rhabdomyosarcoma morphology exhibited the characteristic translocations, including translocation of the FOXO1 gene fusing with the PAX3 or PAX7 gene. No unifying molecular aberrations were identified.

A single-institution retrospective review identified seven cases of malignant ectomesenchymoma.[1] Most patients showed elements of embryonal rhabdomyosarcoma. The mixed neuroectodermal elements were scattered ganglion cells, ganglioneuroma, or ganglioneuroblastoma. Six of seven cases had HRAS variants. The trimethylation at lysine 27 of histone H3 (H3K27me3), typically lost in malignant peripheral nerve sheath tumor, was retained in all cases.

#### Treatment of ectomesenchymoma

Treatment options for ectomesenchymoma include the following:

1. Surgery.
2. Chemotherapy.
3. Radiation therapy.

The Cooperative Weichteilsarkom Studiengruppe (CWS) reported on six patients (aged 0.2–13.5 years) registered over 14 years.[3][Level of evidence C1] The tumors were located in various sites, including the extremities, abdomen, and orbit. All six patients were treated with surgery and chemotherapy directed at rhabdomyosarcoma. Two patients received radiation therapy. Three patients experienced tumor recurrences with rhabdomyosarcoma features. Although data are scant, it appears that the tumor may respond to chemotherapy.[3]

The European paediatric Soft Tissue Sarcoma Study Group (EpSSG) identified ten patients with ectomesenchymoma in a prospectively recorded database.[4] Of the ten cases, seven had an initial local diagnosis of rhabdomyosarcoma. All patients received chemotherapy according to rhabdomyosarcoma strategy, and four patients received radiation therapy. Overall, six patients were alive in first remission, two in second remission, and one after treatment for a second primary cancer. Only the patient with a metastatic tumor at diagnosis died of their disease.

### References

Huang SC, Alaggio R, Sung YS, et al.: Frequent HRAS Mutations in Malignant Ectomesenchymoma: Overlapping Genetic Abnormalities With Embryonal Rhabdomyosarcoma. Am J Surg Pathol 40 (7): 876-85, 2016.26872011
Griffin BB, Chou PM, George D, et al.: Malignant Ectomesenchymoma: Series Analysis of a Histologically and Genetically Heterogeneous Tumor. Int J Surg Pathol 26 (3): 200-212, 2018.28994342
Dantonello TM, Leuschner I, Vokuhl C, et al.: Malignant ectomesenchymoma in children and adolescents: report from the Cooperative Weichteilsarkom Studiengruppe (CWS). Pediatr Blood Cancer 60 (2): 224-9, 2013.22535600
Milano GM, Orbach D, Casanova M, et al.: Malignant ectomesenchymoma in children: The European pediatric Soft tissue sarcoma Study Group experience. Pediatr Blood Cancer 70 (2): e30116, 2023.36440693

## Treatment of Smooth Muscle Tumors

### Leiomyosarcoma Not Otherwise Specified (NOS)

Leiomyosarcoma accounts for 2% of soft tissue sarcomas in patients younger than 20 years (see Table 1).

#### Risk factors

Among 43 children with HIV/AIDS who developed tumors, 8 developed Epstein-Barr virus–associated leiomyosarcoma.[1] Survivors of hereditary retinoblastoma have a statistically significant increased risk of developing leiomyosarcoma, and 78% of these patients were diagnosed 30 or more years after the initial diagnosis of retinoblastoma.[2]

#### Treatment of leiomyosarcoma

There are no standard treatment options for leiomyosarcoma in pediatric patients.

Trabectedin, an alkylating drug with multiple mechanisms of action that damage DNA, has been studied in adults with leiomyosarcoma. There are no studies using trabectedin to treat leiomyosarcoma in pediatric patients.

Results from studies in adult patients include the following:

- In an open-label study of trabectedin in adult patients with recurrent sarcomas, the best overall response rate (complete remission and partial remission) was seen in patients with leiomyosarcoma (7.5%).[3] The clinical benefit rate (included stable disease) was 54% for patients with leiomyosarcoma.
- In another adult study, patients with recurrent liposarcoma and leiomyosarcoma were randomly assigned to receive treatment with either trabectedin or dacarbazine. Patients treated with trabectedin had a 45% reduction in disease progression.[4]
- The French Sarcoma group conducted a randomized trial for the treatment of adult patients with leiomyosarcoma (age range, 52–69 years).[5] Patients were randomly assigned to receive either single-agent doxorubicin (six cycles) or doxorubicin with trabectedin, with continued maintenance therapy using trabectedin for patients in the doxorubicin/trabectedin group who did not have disease progression. Surgery to resect residual disease was allowed in each group after six cycles of therapy. The median overall survival was longer in the doxorubicin/trabectedin group (33 months; 95% confidence interval [CI], 26–48) than in the doxorubicin group (24 months; 95% CI, 19–31). The adjusted hazard ratio for death was 0.65 (95% CI, 0.44–0.95).

### References

Pollock BH, Jenson HB, Leach CT, et al.: Risk factors for pediatric human immunodeficiency virus-related malignancy. JAMA 289 (18): 2393-9, 2003.12746363
Kleinerman RA, Tucker MA, Abramson DH, et al.: Risk of soft tissue sarcomas by individual subtype in survivors of hereditary retinoblastoma. J Natl Cancer Inst 99 (1): 24-31, 2007.17202110
Samuels BL, Chawla S, Patel S, et al.: Clinical outcomes and safety with trabectedin therapy in patients with advanced soft tissue sarcomas following failure of prior chemotherapy: results of a worldwide expanded access program study. Ann Oncol 24 (6): 1703-9, 2013.23385197
Demetri GD, von Mehren M, Jones RL, et al.: Efficacy and Safety of Trabectedin or Dacarbazine for Metastatic Liposarcoma or Leiomyosarcoma After Failure of Conventional Chemotherapy: Results of a Phase III Randomized Multicenter Clinical Trial. J Clin Oncol 34 (8): 786-93, 2016.26371143
Pautier P, Italiano A, Piperno-Neumann S, et al.: Doxorubicin-Trabectedin with Trabectedin Maintenance in Leiomyosarcoma. N Engl J Med 391 (9): 789-799, 2024.39231341

## Treatment of So-Called Fibrohistiocytic Tumors

### Plexiform Fibrohistiocytic Tumor

Plexiform fibrohistiocytic tumor is a rare, low- to intermediate-grade so-called fibrohistiocytic tumor that most commonly affects children and young adults. The median age at presentation ranges from 8 to 14.5 years. However, the tumor has been described in patients as young as 3 months.[1,2]

#### Clinical presentation

The tumor commonly arises as a painless mass in the skin or subcutaneous tissue and most often involves the upper extremities, including the fingers, hand, and wrist.[3-5] Plexiform fibrohistiocytic tumor is an intermediate-grade tumor that rarely metastasizes. However, there are rare reports of the tumor spreading to regional lymph nodes or the lungs.[1,5,6]

#### Genomic alterations

No consistent chromosomal anomalies have been detected, but a t(4;15)(q21;q15) translocation has been reported.[7]

#### Treatment of plexiform fibrohistiocytic tumor

Treatment options for plexiform fibrohistiocytic tumor include the following:

1. Surgery.

Surgery is the treatment of choice, but local recurrence has been reported in 12% to 50% of cases.[8]

### References

Enzinger FM, Zhang RY: Plexiform fibrohistiocytic tumor presenting in children and young adults. An analysis of 65 cases. Am J Surg Pathol 12 (11): 818-26, 1988.2847569
Black J, Coffin CM, Dehner LP: Fibrohistiocytic tumors and related neoplasms in children and adolescents. Pediatr Dev Pathol 15 (1 Suppl): 181-210, 2012.22420728
Moosavi C, Jha P, Fanburg-Smith JC: An update on plexiform fibrohistiocytic tumor and addition of 66 new cases from the Armed Forces Institute of Pathology, in honor of Franz M. Enzinger, MD. Ann Diagn Pathol 11 (5): 313-9, 2007.17870015
Billings SD, Folpe AL: Cutaneous and subcutaneous fibrohistiocytic tumors of intermediate malignancy: an update. Am J Dermatopathol 26 (2): 141-55, 2004.15024197
Remstein ED, Arndt CA, Nascimento AG: Plexiform fibrohistiocytic tumor: clinicopathologic analysis of 22 cases. Am J Surg Pathol 23 (6): 662-70, 1999.10366148
Salomao DR, Nascimento AG: Plexiform fibrohistiocytic tumor with systemic metastases: a case report. Am J Surg Pathol 21 (4): 469-76, 1997.9130995
Redlich GC, Montgomery KD, Allgood GA, et al.: Plexiform fibrohistiocytic tumor with a clonal cytogenetic anomaly. Cancer Genet Cytogenet 108 (2): 141-3, 1999.9973942
Luzar B, Calonje E: Cutaneous fibrohistiocytic tumours - an update. Histopathology 56 (1): 148-65, 2010.20055912

## Treatment of Peripheral Nerve Sheath Tumors

Peripheral nerve sheath tumors have several subtypes, including the following:

- Malignant peripheral nerve sheath tumor (MPNST) not otherwise specified (NOS).
- Malignant triton tumor.

### Malignant Peripheral Nerve Sheath Tumor (MPNST) NOS

MPNSTs account for 5% of soft tissue sarcomas in patients younger than 20 years (see Table 1).

#### Risk factors

MPNST can arise sporadically and in children with neurofibromatosis type 1 (NF1).[1] Among patients with NF1, a family history of MPNST is associated with an increased risk of developing early-onset MPNST.[2]

A rare case of a child with documented neurofibromatosis type 2 (NF2) and a benign neurofibroma had five recurrences of disease. During this time, the lesions progressively lost markers (such as S-100) and acquired clear-cut signs of malignant transformation to MPNST, documented by multiple markers, including the first example of NOTCH2 in this disease.[3]

#### Histological features, diagnostic evaluation, and genomic alterations

The molecular pathogenesis of adult MPNSTs demonstrates inactivating variants in at least three pathways, including NF1, CDKN2A, CDKN2B, and PRC2 complex core components. Similar alterations have been reported in pediatric tumors.[4]

- Inactivating variants of SUZ12 have been described in these tumors and are absent in neurofibromas.[5]
- A DNA methylation array for methylome-based and profile-based chromosomal characterization was performed on 171 peripheral nerve sheath tumors.[6] Atypical neurofibromas and low-grade MPNSTs were indistinguishable, with a common methylation profile and loss of CDKN2A. Epigenomic analysis identified two groups of conventional high-grade MPNSTs sharing a frequent loss of neurofibromin. The larger group showed an additional loss of trimethylation of H3K27me3. The smaller group of patients with predominantly spinal primary sites showed retention of H3K27me3.
- Genomic profiling was performed on 201 MPNSTs.[7] Thirteen of 201 tumors demonstrated BRAF alterations.

The Memorial Sloan Kettering Cancer Center studied archival and consultation material from 64 pediatric and young adult patients (aged 20 years or younger).[4] Fifty-eight percent of patients had a clinical history of NF1. All but one patient had high-grade MPNSTs. Overall, 89% of patients were classified as having high-grade MPNSTs, and 94% of patients had conventional histological features. There were 16 high-grade tumors available for molecular characterization using the MSK-IMPACT assay. These pediatric and adolescent tumors had genomic driver events that were similar to those in adult tumors. The study found genomic perturbations in PRC2 components (SUZ12 or EED; 9 cases), NF1 variants (8 cases), and CDKN2A and CDKN2B deletions (8 cases). Loss of HDK27me3 expression was noted in 82% of conventional high-grade MPNSTs. This finding is a potentially powerful immunohistochemical diagnostic marker for pediatric MPNSTs.

#### Prognostic factors and prognosis

Factors associated with a favorable prognosis include the following:[1,8-10]

- Smaller tumor size. In a multivariate analysis, only tumor size and nuclear TP53 expression were found to be independent predictors of disease-specific survival.[9]
- Male sex.[11]
- Non-Hispanic White race.[11]
- Lower stage.
- Lower histological grade.
- Extremity as the primary site.

Factors associated with an unfavorable prognosis include the following:[12]

- High grade.
- Deep tumor location.
- Locally advanced stage at diagnosis.
- Presence of metastasis at diagnosis. A retrospective review of 140 patients with MPNST from the MD Anderson Cancer Center included children and adolescents. The disease-specific survival at 10 years was 32%. In this series, presence of metastatic disease was associated with a much worse prognosis.[9]
- Macroscopically incomplete resection (R2).
- Inactivation of TP53, either by variant or amplification of MDM2.[13]
- High expression of TP53 and cyclin D1. These markers were identified as adverse prognostic factors using immunohistochemical staining of diagnostic biopsy tissue.[14][Level of evidence C2]

Presence of NF1 appears to be associated with an unfavorable prognosis, but the data are mixed.[4,15]

For patients with localized disease in the MD Anderson Cancer Center study, there was no significant difference in outcome between patients with and without NF1.[9] In other studies, it was not clear whether the absence of NF1 was a favorable prognostic factor as it has been associated with both favorable [8] and unfavorable outcomes.[1,8,10]

In the French Sarcoma Group study, NF1 was associated with other adverse prognostic features, but was not an independent predictor of poor outcome.[12] A retrospective analysis of cancer registry data from the Netherlands identified 784 patients with MPNST; 70 of the patients were aged 18 years or younger.[16][Level of evidence C1] In children with NF1, large tumor size was more common (>5 cm, 92.3% vs. 59.1%). Overall, the estimated 5-year survival rate was 52.4% (standard error [SE], 10.1%) for patients with localized MPNST and NF1, compared with 75.8% (SE, 7.1%) for patients without NF1.

The Cooperative Weichteilsarkom Studiengruppe (CWS) reported a retrospective review of patients with MPNST who were treated on five consecutive CWS trials.[17] A total of 159 patients were analyzed. NF1 was reported in 38 patients (24%). Nodal involvement was documented in 15 patients (9%) at diagnosis, and distant metastases was noted in 15 patients (9%) at diagnosis. Overall, the event-free survival (EFS) rate was 40.5% at 5 years and 36.3% at 10 years. The overall survival (OS) rate was 54.6% at 5 years and 47.1% at 10 years. Older age, positive NF1 status, primary tumor site other than extremity, larger tumor size, higher Intergroup Rhabdomyosarcoma Study (IRS) group, presence of metastatic disease, and failure to achieve first complete remission were identified as adverse prognostic factors for EFS and/or OS in the univariate analysis.

#### Treatment of MPNST

Treatment options for MPNST include the following:

1. Surgery preceded or followed by radiation therapy.[18,19]
2. Chemotherapy, for unresectable tumors.

##### Surgery preceded or followed by radiation therapy

Complete surgical removal of the tumor, whenever possible, is the mainstay of treatment.

The role of radiation therapy is difficult to assess, but durable local control of known postoperative microscopic residual tumor is not ensured after radiation therapy.

##### Chemotherapy

Chemotherapy has achieved objective responses in childhood MPNST.

Evidence (chemotherapy):

1. A large retrospective analysis of the German and Italian experience with this tumor reported the following results:[1]
  - Sixty-five percent of measurable tumors had objective responses to ifosfamide-containing chemotherapy regimens.
  - The analysis did not conclusively demonstrate improved survival with chemotherapy.
  - This retrospective analysis also noted a trend toward improved outcome with postoperative radiation therapy.
2. A series of 37 young patients with MPNST and NF1 showed that most patients had large invasive tumors that were poorly responsive to chemotherapy.[20]
  - The progression-free survival (PFS) rate was 19%, and the 5-year OS rate was 28%.
3. The European paediatric Soft Tissue Sarcoma Study Group (EpSSG) performed a prospective study in patients aged 21 years and younger with MPNST.[21] Surgical resection of primary tumors was classified as R0 if the resection was complete with negative microscopic margins, R1 if the margins were microscopically positive, and R2 if the resection left macroscopic residual tumor. Patients were nonrandomly assigned to one of the following four treatment groups:
  - Cohort 1: Patients with completely resected tumors (R0) who received surgery only (n = 13); the 5-year EFS rate was 92%.
  - Cohort 2: Patients with incompletely resected tumors (R1/R2) who received adjuvant radiation therapy (n = 4); the 5-year EFS rate was 33%.
  - Cohort 3: Patients with incompletely resected tumors (R1/R2) who received adjuvant chemotherapy (n = 7); the 5-year EFS rate was 29%.
  - Cohort 4: Patients who received either chemotherapy before surgical resection and/or who had nodal involvement (n = 27); the 5-year EFS rate was 52%.
  For patients who received chemotherapy, treatment consisted of four courses of ifosfamide/doxorubicin and two courses of ifosfamide concomitant with radiation therapy (50.4–54 Gy).
  - The response rate to chemotherapy (partial response + complete response) in patients with measurable disease was 46%.
  - The presence of NF1 (51% of patients) was an independent poor prognostic factor for OS and EFS.
4. In a study of pediatric and adult patients with either sporadic (n = 14) or chemotherapy-naïve, NF1-associated (n = 34) MPNST, patients were treated with two cycles of ifosfamide and doxorubicin and two cycles of ifosfamide and etoposide.[22]
  - Response rates were lower in patients with NF1-associated tumors than in patients with sporadic tumors (17.9% vs. 44.4%). However, the premature closure of the study did not allow sufficient power to detect meaningful differences in objective responses between the two groups.
  - The rates of stable disease were similar between the two groups.

#### Recurrent MPNST

Of 120 patients enrolled in Italian pediatric protocols from 1979 to 2004, an analysis identified 73 patients younger than 21 years with relapsed MPNST. Treatment options included surgery, radiation therapy, and chemotherapy.[23]

- The time to relapse from initial diagnosis ranged from 1 month to 204 months, with a median time to relapse of 7 months.
- Median OS from first relapse was 11 months, with an OS rate of 39% at 1 year and 16% at 5 years.
- The factors associated with a higher probability of survival after relapse were lower tumor invasiveness at initial presentation, longer time to relapse, and complete surgical resection of the tumor at relapse.

A retrospective study evaluated nine patients with unresectable or metastatic MPNST (seven patients were previously treated) who were treated with selinexor with or without doxorubicin. Three patients experienced a partial response that lasted for 3 months to longer than 8 months, and four patients had stable disease.[24]

#### Treatment options under clinical evaluation

Information about National Cancer Institute (NCI)-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- NCT04465643 (https://www.cancer.gov/clinicaltrials/NCT04465643) (Neoadjuvant Nivolumab Plus Ipilimumab for Newly Diagnosed Malignant Peripheral Nerve Sheath Tumor): The purpose of the study is to evaluate the safety and feasibility of neoadjuvant nivolumab plus ipilimumab before standard therapy (surgery, chemotherapy, or radiation therapy) in patients with NF1 and newly diagnosed premalignant and malignant peripheral nerve sheath tumors for whom surgery for resection of tumor is indicated.

### Malignant Triton Tumor

Malignant triton tumors are now classified as a variant of MPNSTs. They occur most often in patients with NF1 and consist of neurogenic and rhabdomyoblastic components.[25] Most malignant triton tumors are reported in adults, although they may also arise in children and adolescents.[26]

Distinguishing between malignant triton tumors and NF1-altered rhabdomyosarcomas can be difficult. The genomic characteristics of malignant triton tumors can aid in differentiating between the two tumors. CDKN2A deep deletions and loss-of-function alterations in genes of the PRC2 complex (e.g., SUZ12 and EED1) are commonly observed in malignant triton tumors, while they are uncommon in NF1-altered rhabdomyosarcomas. The loss of PRC2 function leads to loss of H3K27me3 expression, a finding that is common in malignant triton tumors. H3K27me3 expression is generally maintained in rhabdomyosarcomas.[26-28]

### References

Carli M, Ferrari A, Mattke A, et al.: Pediatric malignant peripheral nerve sheath tumor: the Italian and German soft tissue sarcoma cooperative group. J Clin Oncol 23 (33): 8422-30, 2005.16293873
Malbari F, Spira M, B Knight P, et al.: Malignant Peripheral Nerve Sheath Tumors in Neurofibromatosis: Impact of Family History. J Pediatr Hematol Oncol 40 (6): e359-e363, 2018.29683959
Agresta L, Salloum R, Hummel TR, et al.: Malignant peripheral nerve sheath tumor: Transformation in a patient with neurofibromatosis type 2. Pediatr Blood Cancer 66 (2): e27520, 2019.30408304
Agaram NP, Wexler LH, Chi P, et al.: Malignant peripheral nerve sheath tumor in children: A clinicopathologic and molecular study with parallels to the adult counterpart. Genes Chromosomes Cancer 62 (3): 131-138, 2023.36414547
Zhang M, Wang Y, Jones S, et al.: Somatic mutations of SUZ12 in malignant peripheral nerve sheath tumors. Nat Genet 46 (11): 1170-2, 2014.25305755
Röhrich M, Koelsche C, Schrimpf D, et al.: Methylation-based classification of benign and malignant peripheral nerve sheath tumors. Acta Neuropathol 131 (6): 877-87, 2016.26857854
Kaplan HG, Rostad S, Ross JS, et al.: Genomic Profiling in Patients With Malignant Peripheral Nerve Sheath Tumors Reveals Multiple Pathways With Targetable Mutations. J Natl Compr Canc Netw 16 (8): 967-974, 2018.30099373
Hagel C, Zils U, Peiper M, et al.: Histopathology and clinical outcome of NF1-associated vs. sporadic malignant peripheral nerve sheath tumors. J Neurooncol 82 (2): 187-92, 2007.17111191
Zou C, Smith KD, Liu J, et al.: Clinical, pathological, and molecular variables predictive of malignant peripheral nerve sheath tumor outcome. Ann Surg 249 (6): 1014-22, 2009.19474676
Okada K, Hasegawa T, Tajino T, et al.: Clinical relevance of pathological grades of malignant peripheral nerve sheath tumor: a multi-institution TMTS study of 56 cases in Northern Japan. Ann Surg Oncol 14 (2): 597-604, 2007.17103076
Amirian ES, Goodman JC, New P, et al.: Pediatric and adult malignant peripheral nerve sheath tumors: an analysis of data from the surveillance, epidemiology, and end results program. J Neurooncol 116 (3): 609-16, 2014.24390465
Valentin T, Le Cesne A, Ray-Coquard I, et al.: Management and prognosis of malignant peripheral nerve sheath tumors: The experience of the French Sarcoma Group (GSF-GETO). Eur J Cancer 56: 77-84, 2016.26824706
Høland M, Kolberg M, Danielsen SA, et al.: Inferior survival for patients with malignant peripheral nerve sheath tumors defined by aberrant TP53. Mod Pathol 31 (11): 1694-1707, 2018.29946184
Krawczyk MA, Karpinsky G, Izycka-Swieszewska E, et al.: Immunohistochemical assessment of cyclin D1 and p53 is associated with survival in childhood malignant peripheral nerve sheath tumor. Cancer Biomark 24 (3): 351-361, 2019.30883338
Akshintala S, Mallory NC, Lu Y, et al.: Outcome of Patients With Malignant Peripheral Nerve Sheath Tumors Enrolled on Sarcoma Alliance for Research Through Collaboration (SARC) Phase II Trials. Oncologist 28 (5): 453-459, 2023.36724001
Martin E, Coert JH, Flucke UE, et al.: Neurofibromatosis-associated malignant peripheral nerve sheath tumors in children have a worse prognosis: A nationwide cohort study. Pediatr Blood Cancer 67 (4): e28138, 2020.31889416
Meister MT, Scheer M, Hallmen E, et al.: Malignant peripheral nerve sheath tumors in children, adolescents, and young adults: Treatment results of five Cooperative Weichteilsarkom Studiengruppe (CWS) trials and one registry. J Surg Oncol 122 (7): 1337-1347, 2020.32812260
Bahig H, Roberge D, Bosch W, et al.: Agreement among RTOG sarcoma radiation oncologists in contouring suspicious peritumoral edema for preoperative radiation therapy of soft tissue sarcoma of the extremity. Int J Radiat Oncol Biol Phys 86 (2): 298-303, 2013.23474110
Baldini EH, Wang D, Haas RL, et al.: Treatment Guidelines for Preoperative Radiation Therapy for Retroperitoneal Sarcoma: Preliminary Consensus of an International Expert Panel. Int J Radiat Oncol Biol Phys 92 (3): 602-12, 2015.26068493
Ferrari A, Bisogno G, Macaluso A, et al.: Soft-tissue sarcomas in children and adolescents with neurofibromatosis type 1. Cancer 109 (7): 1406-12, 2007.17330850
van Noesel MM, Orbach D, Brennan B, et al.: Outcome and prognostic factors in pediatric malignant peripheral nerve sheath tumors: An analysis of the European Pediatric Soft Tissue Sarcoma Group (EpSSG) NRSTS-2005 prospective study. Pediatr Blood Cancer 66 (10): e27833, 2019.31241238
Higham CS, Steinberg SM, Dombi E, et al.: SARC006: Phase II Trial of Chemotherapy in Sporadic and Neurofibromatosis Type 1 Associated Chemotherapy-Naive Malignant Peripheral Nerve Sheath Tumors. Sarcoma 2017: 8685638, 2017.29138631
Bergamaschi L, Bisogno G, Manzitti C, et al.: Salvage rates and prognostic factors after relapse in children and adolescents with malignant peripheral nerve sheath tumors. Pediatr Blood Cancer 65 (2): , 2018.28926683
Al-Ezzi E, Gounder M, Watson G, et al.: Selinexor, a First in Class, Nuclear Export Inhibitor for the Treatment of Advanced Malignant Peripheral Nerve Sheath Tumor. Oncologist 26 (4): e710-e714, 2021.33512749
WHO Classification of Tumours Editorial Board: WHO Classification of Tumours. Volume 3: Soft Tissue and Bone Tumours. 5th ed., IARC Press, 2020.
de Traux de Wardin H, Dermawan JK, Vanoli F, et al.: NF1-Driven Rhabdomyosarcoma Phenotypes: A Comparative Clinical and Molecular Study of NF1-Mutant Rhabdomyosarcoma and NF1-Associated Malignant Triton Tumor. JCO Precis Oncol 8: e2300597, 2024.38603649
Schaefer IM, Fletcher CD, Hornick JL: Loss of H3K27 trimethylation distinguishes malignant peripheral nerve sheath tumors from histologic mimics. Mod Pathol 29 (1): 4-13, 2016.26585554
Hornick JL, Nielsen GP: Beyond "Triton": Malignant Peripheral Nerve Sheath Tumors With Complete Heterologous Rhabdomyoblastic Differentiation Mimicking Spindle Cell Rhabdomyosarcoma. Am J Surg Pathol 43 (10): 1323-1330, 2019.31107719

## Treatment of Pericytic (Perivascular) Tumors

Pericytic (perivascular) tumors have several subtypes, including the following:

- Myopericytoma.
- Infantile myofibromatosis.

### Myopericytoma

Infantile hemangiopericytoma, a subtype of myopericytoma, is a highly vascularized tumor of uncertain origin.

For children with hemangiopericytomas, those younger than 1 year seem to have a better prognosis than children older than 1 year.[1-3]

#### Histology

Histologically, hemangiopericytomas are composed of packed round or fusiform cells that are arranged around a complex vasculature, forming many branch-like structures. Hyalinization is often present. Infantile hemangiopericytomas have similar histology but many are multilobular with vasculature outside the tumor mass.[4]

#### Treatment and outcome of infantile hemangiopericytomas

Treatment options for infantile hemangiopericytomas include the following:

1. Chemotherapy.

Evidence (chemotherapy):

1. In a series of 17 children, the differences in metastatic potential and response to treatment were clearly demonstrated for adult and infantile hemangiopericytomas. Eleven children were older than 1 year. Several of these patients had disease in the lymph nodes or lungs.[5]
  - Three patients with stage I disease survived, although one patient had recurrence in the lungs.
  - Eight patients had stage II or stage III disease. Two of these patients survived and six patients had disease progression and died.
  - Six patients had infantile hemangiopericytoma, five of which were greater than stage I. All six patients survived, and three patients had good responses to vincristine, actinomycin, and cyclophosphamide.

Several studies have reported on soft tissue sarcomas in children that were more akin to infantile myofibromatosis or hemangiopericytoma.[6,7] Rather than the ETV6::NTRK3 fusion protein seen in congenital infantile fibrosarcoma, a LMNA::NTRK1 fusion protein was identified.[8] One patient carrying this fusion responded to crizotinib. For more information about infantile myofibromatosis, see the Infantile Myofibromatosis section.

### Infantile Myofibromatosis

Infantile myofibromatosis is a fibrous tumor of infancy and childhood that most commonly presents in the first 2 years of life.[9]

The lesion can present as a single subcutaneous nodule (myofibroma) most commonly involving the head and neck region, or lesions can affect multiple skin areas, muscle, and bone (myofibromatosis).[10-13]

#### Genomic alterations and genetic testing

Somatic gain-of-function PDGFRB variants have been identified in sporadic cases of infantile myofibromatosis, including activating single nucleotide variants and in-frame indels and duplications.[14,15] PDGFRB variants are observed in most cases with multicentric nodules, but are less common in cases with solitary myofibroma.[15,16] Some PDGFRB variants that cause infantile myofibromatosis are sensitive to tyrosine kinase inhibitors like imatinib.[15,16]

An inherited autosomal dominant form of infantile myofibromatosis has been described. It is associated with germline pathogenic variants of the PDGFRB gene, with the R561C variant being most commonly observed.[17-19] The R561C variant is a relatively weak activator of PDGFRB, which may explain the presence of additional PDGFRB variants with stronger activity in some familial infantile myofibromatosis cases.[16,17]

The European Society for Paediatric Oncology Host Genome Working Group developed counseling and germline testing guidelines for these groups of children. This group recommends germline analysis for children with infantile myofibromatosis who have at least one of the following criteria:[20]

- Multicentric disease.
- First- or second-degree relatives with infantile myofibromatosis or soft tissue nodules during childhood.
- A known PDGFRB germline pathogenic variant in the family.
- Suspected germline mosaic PDGFRB pathogenic variants.

#### Treatment and outcome of infantile myofibromatosis

Patients with these tumors usually have an excellent prognosis and the tumors can regress spontaneously. However, about one-third of cases with multicentric involvement will also have visceral involvement, and the prognosis for these patients is poor.[12,13,21]

Treatment options for infantile myofibromatosis include the following:

1. Observation.
2. Chemotherapy.
3. Tyrosine kinase inhibitors effective against PDGFRB.

Ninety-five patients were prospectively enrolled in five Cooperative Weichteilsarkom Studiengruppe (CWS) trials and one registry trial between 1981 and 2016.[22] Localized disease was diagnosed in 71 patients. Forty-two (59%) of these patients were infants younger than 12 months. The mainstay of treatment (applied to 55 children) was watch and wait after initial biopsy or resection. Systemic therapy was only recommended in cases of life-threatening progressive disease or in cases of compression of vital structures or organ dysfunction in the setting of progressive disease. Based on these criteria, chemotherapy was administered to 16 of 71 patients as an individual decision at the treating center: 8 patients received methotrexate/vinblastine, 5 patients received vincristine/dactinomycin/cyclophosphamide (VAC), and 3 patients received other therapies.

- Of the patients who received chemotherapy, nine could be assessed for response. Two patients experienced a complete remission (CR) or partial remission (PR) (objective response rate, 22%).
- Overall, 77 patients were alive in CR, and 10 patients were alive in PR. Three patients died of progressive disease.
- The 5-year event-free survival (EFS) rate was 73% for patients with localized disease and 51% for patients with multifocal disease.
- The 5-year overall survival (OS) rate was 95% for patients with localized or multifocal disease.

The use of combination chemotherapy with vincristine/dactinomycin and vinblastine/methotrexate have proven effective in cases of multicentric disease with visceral involvement and in cases in which the disease has progressed and has threatened the life of the patient (e.g., upper airway obstruction).[12,13,23]

Case reports have described prompt tumor regression in patients with infantile myofibromatosis that have PDGFRB variants when treated with tyrosine kinase inhibitors like imatinib and sunitinib, which inhibit the PDGFRB gain-of-function variant in the tumor.[24-27]

### References

Rodriguez-Galindo C, Ramsey K, Jenkins JJ, et al.: Hemangiopericytoma in children and infants. Cancer 88 (1): 198-204, 2000.10618624
Ferrari A, Casanova M, Bisogno G, et al.: Hemangiopericytoma in pediatric ages: a report from the Italian and German Soft Tissue Sarcoma Cooperative Group. Cancer 92 (10): 2692-8, 2001.11745205 21610147
Bien E, Stachowicz-Stencel T, Godzinski J, et al.: Retrospective multi-institutional study on hemangiopericytoma in Polish children. Pediatr Int 51 (1): 19-24, 2009.19371273
Weiss SW, Goldblum JR: Enzinger and Weiss's Soft Tissue Tumors. 5th ed. Mosby, 2008.
Fernandez-Pineda I, Parida L, Jenkins JJ, et al.: Childhood hemangiopericytoma: review of St Jude Children's Research Hospital. J Pediatr Hematol Oncol 33 (5): 356-9, 2011.21602721
Haller F, Knopf J, Ackermann A, et al.: Paediatric and adult soft tissue sarcomas with NTRK1 gene fusions: a subset of spindle cell sarcomas unified by a prominent myopericytic/haemangiopericytic pattern. J Pathol 238 (5): 700-10, 2016.26863915
Wong V, Pavlick D, Brennan T, et al.: Evaluation of a Congenital Infantile Fibrosarcoma by Comprehensive Genomic Profiling Reveals an LMNA-NTRK1 Gene Fusion Responsive to Crizotinib. J Natl Cancer Inst 108 (1): , 2016.26563356
Doebele RC, Davis LE, Vaishnavi A, et al.: An Oncogenic NTRK Fusion in a Patient with Soft-Tissue Sarcoma with Response to the Tropomyosin-Related Kinase Inhibitor LOXO-101. Cancer Discov 5 (10): 1049-57, 2015.26216294
Wiswell TE, Davis J, Cunningham BE, et al.: Infantile myofibromatosis: the most common fibrous tumor of infancy. J Pediatr Surg 23 (4): 315-8, 1988.3385581
Chung EB, Enzinger FM: Infantile myofibromatosis. Cancer 48 (8): 1807-18, 1981.7284977
Modi N: Congenital generalised fibromatosis. Arch Dis Child 57 (11): 881-2, 1982.7149764
Levine E, Fréneaux P, Schleiermacher G, et al.: Risk-adapted therapy for infantile myofibromatosis in children. Pediatr Blood Cancer 59 (1): 115-20, 2012.22038698
Larralde M, Hoffner MV, Boggio P, et al.: Infantile myofibromatosis: report of nine patients. Pediatr Dermatol 27 (1): 29-33, 2010 Jan-Feb.20199406
Agaimy A, Bieg M, Michal M, et al.: Recurrent Somatic PDGFRB Mutations in Sporadic Infantile/Solitary Adult Myofibromas But Not in Angioleiomyomas and Myopericytomas. Am J Surg Pathol 41 (2): 195-203, 2017.27776010
Arts FA, Sciot R, Brichard B, et al.: PDGFRB gain-of-function mutations in sporadic infantile myofibromatosis. Hum Mol Genet 26 (10): 1801-1810, 2017.28334876
Dachy G, de Krijger RR, Fraitag S, et al.: Association of PDGFRB Mutations With Pediatric Myofibroma and Myofibromatosis. JAMA Dermatol 155 (8): 946-950, 2019.31017643
Cheung YH, Gayden T, Campeau PM, et al.: A recurrent PDGFRB mutation causes familial infantile myofibromatosis. Am J Hum Genet 92 (6): 996-1000, 2013.23731537
Martignetti JA, Tian L, Li D, et al.: Mutations in PDGFRB cause autosomal-dominant infantile myofibromatosis. Am J Hum Genet 92 (6): 1001-7, 2013.23731542
Murray N, Hanna B, Graf N, et al.: The spectrum of infantile myofibromatosis includes both non-penetrance and adult recurrence. Eur J Med Genet 60 (7): 353-358, 2017.28286173
Hettmer S, Dachy G, Seitz G, et al.: Genetic testing and surveillance in infantile myofibromatosis: a report from the SIOPE Host Genome Working Group. Fam Cancer 20 (4): 327-336, 2021.32888134
Gopal M, Chahal G, Al-Rifai Z, et al.: Infantile myofibromatosis. Pediatr Surg Int 24 (3): 287-91, 2008.18074145
Sparber-Sauer M, Vokuhl C, Seitz G, et al.: Infantile myofibromatosis: Excellent prognosis but also rare fatal progressive disease. Treatment results of five Cooperative Weichteilsarkom Studiengruppe (CWS) trials and one registry. Pediatr Blood Cancer 69 (3): e29403, 2022.34636137
Weaver MS, Navid F, Huppmann A, et al.: Vincristine and Dactinomycin in Infantile Myofibromatosis With a Review of Treatment Options. J Pediatr Hematol Oncol 37 (3): 237-41, 2015.25389917
Weller JM, Keil VC, Gielen GH, et al.: PDGRFB mutation-associated myofibromatosis: Response to targeted therapy with imatinib. Am J Med Genet A 179 (9): 1895-1897, 2019.31291054
Wenger TL, Bly RA, Wu N, et al.: Activating variants in PDGFRB result in a spectrum of disorders responsive to imatinib monotherapy. Am J Med Genet A 182 (7): 1576-1591, 2020.32500973
Mudry P, Slaby O, Neradil J, et al.: Case report: rapid and durable response to PDGFR targeted therapy in a child with refractory multiple infantile myofibromatosis and a heterozygous germline mutation of the PDGFRB gene. BMC Cancer 17 (1): 119, 2017.28183292
Pond D, Arts FA, Mendelsohn NJ, et al.: A patient with germ-line gain-of-function PDGFRB p.N666H mutation and marked clinical response to imatinib. Genet Med 20 (1): 142-150, 2018.28726812

## Treatment of Tumors of Uncertain Differentiation

Tumors of uncertain differentiation have many subtypes, including the following:

- Myxoma not otherwise specified (NOS) (benign).
- Synovial sarcoma NOS (poorly differentiated, spindle cell, and biphasic varieties).
- Epithelioid sarcoma.
- Alveolar soft part sarcoma.
- Clear cell sarcoma NOS.
- Extraskeletal myxoid chondrosarcoma.
- Desmoplastic small round cell tumor.
- Rhabdoid tumor NOS (extrarenal).
- Perivascular epithelioid tumor (PEComa), malignant.
- Undifferentiated sarcoma.
- Pleomorphic sarcoma, undifferentiated.
- Intracranial mesenchymal tumor.
- Round cell sarcoma, undifferentiated.

### Myxoma NOS

#### Carney complex

Carney complex is an autosomal dominant syndrome caused by variants in the PRKAR1A gene, located on chromosome 17.[1] The syndrome is characterized by cardiac and cutaneous myxomas, pale brown to brown lentigines, blue nevi, primary pigmented nodular adrenocortical disease causing Cushing syndrome, and a variety of endocrine and nonendocrine tumors, including pituitary adenomas, thyroid tumors, and large cell calcifying Sertoli cell tumor of the testis.[1-3] There are published surveillance guidelines (https://www.ncbi.nlm.nih.gov/books/NBK1286/) for patients with Carney complex that include cardiac, testicular, and thyroid ultrasonography.

For patients with the Carney complex, prognosis depends on the frequency of recurrences of cardiac and skin myxomas and other tumors.

For more information about the treatment of conditions related to Carney complex, see the following summaries:

- Childhood Cardiac Tumors Treatment.
- Childhood Testicular Cancer Treatment.
- Childhood Thyroid Cancer Treatment.

### Synovial Sarcoma NOS (Poorly Differentiated, Spindle Cell, and Biphasic Varieties)

Synovial sarcoma accounts for 9% of soft tissue sarcomas in patients younger than 20 years (see Table 1).

Synovial sarcoma is one of the most common nonrhabdomyosarcomatous soft tissue sarcoma (NRSTS) in children and adolescents. In a review of the Surveillance, Epidemiology, and End Results (SEER) Program database from 1973 to 2005, 1,268 patients with synovial sarcoma were identified. Approximately 17% of these patients were children and adolescents, and the median age at diagnosis was 34 years.[4] In addition, in the Children's Oncology Group (COG) ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) and European paediatric Soft Tissue Sarcoma Study Group (EpSSG) 2005 protocols, synovial sarcoma was the single most common histological subtype.[5]

#### Clinical presentation

The most common primary tumor location is the extremities, followed by trunk and head and neck.[4] Rarely, a synovial sarcoma may arise in the heart or pericardium or appear with a pleuropulmonary presentation.[6-9]

The most common site of metastasis is the lung.[10,11] The risk of metastases is highly influenced by tumor size. Patients with tumors that are larger than 5 cm have an estimated 32-fold higher risk of developing metastases compared with patients who have tumors smaller than 5 cm.

The Cooperative Weichteilsarkom Studiengruppe (CWS) reported on 432 patients younger than 21 years diagnosed with synovial sarcoma between 1981 and 2018.[12] The study compared three age groups of patients: children (aged 0–12 years; n = 176), adolescents (aged 13–16 years; n = 178), and young adults (aged 17–21 years; n = 78).

- The proportion of invasive tumors was significantly higher in older patients (children, 33%; adolescents, 39%; and young adults, 54%; P = .009).
- The proportion of tumors larger than 10 cm (children, 13%; adolescents, 21%; and young adults, 31%; P = .006) and the presence of metastasis at first diagnosis were also higher in older patients (children, 6%; adolescents, 10%; and young adults, 21%; P = .001).

#### Histological features, diagnostic evaluation, and genomic alterations

Synovial sarcoma can be subclassified as the following types:

- Synovial sarcoma, spindle cell.
- Synovial sarcoma, biphasic.
- Synovial sarcoma, poorly differentiated.

The diagnosis of synovial sarcoma is made by immunohistochemical analysis, ultrastructural findings, and demonstration of the specific chromosomal translocation t(x;18)(p11.2;q11.2). This abnormality is specific for synovial sarcoma and is found in all morphological subtypes. Synovial sarcoma results in rearrangement of the SS18 gene on chromosome 18 with one of the subtypes (1, 2, or 4) of the SSX gene on chromosome X.[13,14] It is thought that the SS18::SSX fusion transcript promotes epigenetic silencing of key tumor suppressor genes.[15]

In one report, reduced SMARCB1 nuclear reactivity on immunohistochemical staining was seen in 49 cases of synovial sarcoma, suggesting that this pattern may help distinguish synovial sarcoma from other histologies.[16]

#### Prognostic factors

Favorable prognostic factors

Patients younger than 10 years have more favorable outcomes and clinical features than older patients.

Favorable clinical features include the following:[4,17-19]

- Extremity primary tumors.
- Smaller tumors.
- Localized disease.
- Response to chemotherapy was correlated with improved survival in one meta-analysis.

Unfavorable prognostic factors

The following studies have reported multiple factors associated with unfavorable outcomes:

- In a retrospective analysis of synovial sarcoma in children and adolescents who were treated in Germany and Italy, tumor size (>5 cm or ≤5 cm in greatest dimension) was an important predictor of event-free survival (EFS).[20] In this analysis, local invasiveness conferred an inferior probability of EFS, but surgical margins were not associated with clinical outcome.
- In a single-institution retrospective analysis of 111 patients with synovial sarcoma who were younger than 22 years at diagnosis, larger tumor size, greater depth in tissue, greater local invasiveness, and more proximal tumor location were associated with poorer overall survival (OS).[21][Level of evidence C1]
- A multicenter analysis included 219 children from various treating centers, including Germany, St. Jude Children's Research Hospital (SJCRH), Instituto Tumori, and MD Anderson Cancer Center. The study reported an estimated 5-year OS rate of 80% and an EFS rate of 72%.[19] In this analysis, an interaction between tumor size and invasiveness was observed. In multivariate analysis, patients with large or invasive tumors or with Intergroup Rhabdomyosarcoma Study (IRS) group III disease (localized, incompletely resected or with biopsy only) and group IV disease (metastases at diagnosis) had decreased OS. Treatment with radiation therapy was related to improved OS (hazard ratio [HR], 0.4; 95% confidence interval [CI], 0.2–0.7). In patients with IRS group III disease, objective response to chemotherapy (18 of 30 [60%]) correlated with improved survival.
- Expression and genomic index prognostic signatures have been studied in synovial sarcoma. Complex genomic profiles, with greater rearrangement of the genome, are more common in adults than in younger patients with synovial sarcoma and are associated with a higher risk of metastasis.[22]
- A review of 84 patients with localized synovial sarcoma who had information on fusion status (SS18::SSX) and histological grading found no difference in OS according to these criteria. However, for tumor size at diagnosis, the study showed that patients with tumors between 5 cm and 10 cm had a worse prognosis than those with smaller tumors (P = .02). Patients with tumors larger than 10 cm had an even worse OS (P = .0003).[23][Level of evidence C1]
- The German CWS group reviewed 27 evaluable patients younger than 21 years with pulmonary metastases among 296 patients with synovial sarcoma. All patients had metastasis to the lungs. The 5-year EFS rate was 26%, and the OS rate was 30%. The most important prognostic factor at presentation was that the metastases were limited to one lesion in one lung or one lesion in both lungs (a group they termed oligometastatic). Treatment elements associated with superior survival were adequate local therapy of the primary tumor and, if feasible, for the metastases. The use of whole-lung irradiation did not correlate with better outcomes.[24][Level of evidence C1]
- The EpSSG designed a genomic index for synovial sarcoma.[25][Level of evidence C2] Genomic index was defined as A^2^/C, where A is the total number of alterations (segmental gains and losses) and C is the number of involved chromosomes on array comparative genomic hybridization results. In a multivariate analysis of 61 pediatric, adolescent, and young adult patients (aged <25 years), high genomic index was an independent predictor of decreased EFS and OS.
- In adults, factors such as International Union Against Cancer/American Joint Committee on Cancer stage III and stage IVA, poor tumor necrosis, truncal location, elevated mitotic rate, older age, and higher histological grade have been associated with a worse prognosis.[26-28]

#### Treatment of synovial sarcoma

Treatment options for synovial sarcoma include the following:

1. Surgery alone.
2. Surgery and chemotherapy, with or without radiation therapy.[29,30]

##### Surgery alone

Evidence (surgery alone):

1. The COG and the EpSSG reported a combined analysis of 60 patients younger than 21 years with localized synovial sarcoma prospectively assigned to surgery without adjuvant radiation therapy or chemotherapy.[31] Enrollment was limited to patients with initial complete resection with histologically free margins, with a grade 2 tumor of any size or a grade 3 tumor 5 cm or smaller.
  - The 3-year EFS rate was 90% (median follow-up, 5.2 years; range, 1.9–9.1 years).
  - All eight events were local tumor recurrence; no metastatic recurrences were seen.
  - All patients with recurrent disease were effectively treated with second-line therapy, resulting in an OS rate of 100%.
  - Therefore, the authors concluded that a surgery-only approach was optimal for patients who achieved an R0 resection (complete resection with negative microscopic margins) and had tumors smaller than 5 cm, regardless of grade.

##### Surgery and chemotherapy, with or without radiation therapy

Synovial sarcoma appears to be more sensitive to chemotherapy than many other soft tissue sarcomas. Children with synovial sarcoma seem to have a better prognosis than adults with synovial sarcoma.[11,28,32-37]

The most commonly used chemotherapy regimens for the treatment of synovial sarcoma incorporate ifosfamide and doxorubicin.[19,35,38] Response rates to the ifosfamide and doxorubicin regimen are higher than in other NRSTS.[39]

Evidence (surgery and chemotherapy with or without radiation therapy):

1. Several treatment centers advocate chemotherapy after resection and radiation therapy for children and young adults with synovial sarcoma.[19,20,40-42]
2. The International Society of Pediatric Oncology-Malignant Mesenchymal Tumors studies showed that select patients (young age, <5 cm resected tumors) with nonmetastatic synovial sarcoma treated with chemotherapy can have excellent outcomes in the absence of radiation therapy. However, it is still unclear whether that approach obviates an advantage of radiation for local or regional control.[41]
3. A German trial suggested a benefit for postoperative chemotherapy in children with synovial sarcoma.[42]
4. A meta-analysis also suggested that chemotherapy may provide benefit.[19]
5. The COG reported an analysis of the subset of patients with synovial sarcoma treated on the ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) trial. This was a prospective treatment assignment trial for patients younger than 30 years with NRSTS.[43] They analyzed the outcomes of 138 eligible patients.
  - Overall, R0 resection or R1 resection (microscopically positive margins) of the primary tumor was achieved in 129 patients (93.5%): 69 patients (53.5%) at study entry and 60 patients (46.5%) after neoadjuvant chemotherapy. Of these, 104 patients (80.6%) had an R0 resection: 55 patients (53%) at study entry and 49 patients (47%) after neoadjuvant chemotherapy.
  - In the 60 patients who received neoadjuvant chemotherapy, response was evaluable in 55 patients. Two patients (3.6%) had complete responses, 9 (16.4%) had partial responses, 41 (74.6%) had stable disease, and 3 (5.5%) had progressive disease. The tissue from 57 tumors was centrally reviewed after definitive resection. Forty-one tumors (72%) had less than 90% necrosis, and 16 tumors (28%) had 90% necrosis or more.
  - The study prospectively defined three risk groups:
    - Low risk (about 50% of population): Patients with nonmetastatic, grossly resected tumors, except patients who had tumors that were both high grade and >5 cm in maximal diameter.
    - Intermediate risk (about 35% of population): Patients with nonmetastatic tumors that were both high grade and >5 cm in maximal diameter and patients with nonmetastatic, nonresectable tumors regardless of grade and size.
    - High risk (about 15% of population): Patients with metastatic tumors, including those with metastases restricted to regional lymph nodes.
  - For the 46 patients in the low-risk group, the 5-year EFS rate was 81.9% (95% CI, 69%–94.8%), and the OS rate was 97.7% (95% CI, 92.7%–100%).
  - For the 23 patients in the intermediate-risk group (treatment arm C), the 5-year EFS rate was 64% (95% CI, 42.4%–85.8%), and the OS rate was 89.5% (95% CI, 75.3%–100%).
  - For the 49 patients in the intermediate-risk group (treatment arm D), the 5-year EFS rate was 71.2% (95% CI, 56.5%–85.9%), and the OS rate was 86.5% (95% CI, 75.6%–97.3%).
  - For the 21 patients in the high-risk group, the 5-year EFS rate was 7.6% (95% CI, 0%–22%), and the OS rate was 12.5% (95% CI, 0%–28.7%).
6. The EpSSG performed a prospective study of patients younger than 21 years with synovial sarcoma (CCLG-EPSSG-NRSTS-2005 [NCT00334854 (https://www.cancer.gov/clinicaltrials/NCT00334854)]).[44][Level of evidence C1] Patients were stratified into the following three risk groups and nonrandomly assigned to treatment by risk group:
  - Low-risk patients had IRS group I tumors less than 5 cm in size and nonaxial primary tumors.
  - Intermediate-risk patients had no axial primary tumors and IRS group I tumors greater than 5 cm or IRS group II tumors.
  - High-risk patients included all patients with axial primary sites (head and neck, lung and pleura, trunk, retroperitoneal), IRS group III tumors, or N1 tumors.
  Outcomes for patients treated on the CCLG-EPSSG-NRSTS-2005 trial are described in Table 12.
  Table 12. Event-Free Survival (EFS) and Overall Survival (OS) in Patients With Low-, Intermediate-, and High-Risk Synovial Sarcoma Treated on the CCLG-EPSSG-NRSTS-2005 Trial
  Risk Group | Treatment | 3-Year EFS Rate (%) | 3-Year OS Rate (%)
  Low | Surgery alone | 92 | 100
  Intermediate | Surgery, 3–6 cycles chemotherapy^a^, ± RT^b^ | 91 | 100
  High (IRS group III) | 3 cycles of chemotherapy^a^, surgery, 3 additional cycles of chemotherapy, ± RT^b^ | 77 | 94
  High (axial primary sites) | Surgery, 6 cycles of chemotherapy^a^, RT^b^ | 78 | 100
  IRS = Intergroup Rhabdomyosarcoma Study; RT = radiation therapy.
  ^a^Chemotherapy was ifosfamide/doxorubicin, with doxorubicin omitted during radiation therapy.
  ^b^59.4 Gy in cases without the option of secondary resection; 50.4 Gy as preoperative radiation therapy; 50.4, 54, and 59.4 Gy as postoperative radiation therapy, in the case of R0, R1, and R2 resections, respectively (no additional radiation therapy in the case of secondary complete resections with free margins, in children younger than 6 years).
7. The CWS reported results from a prospective trial for the treatment of patients with synovial sarcoma. Eligibility was restricted to patients with localized tumors with macroscopic residual disease after first surgery, before the initiation of systemic therapy (IRS III) and no clinically detectable metastatic disease. There were 145 patients in the study with a median age of 14.5 years (range, 0.2–33.2 years). The protocols recommended but did not require radiation therapy to be given before definitive tumor resection. Radiation therapy was administered to 115 patients (79%), and 23 patients did not receive radiation therapy (no information documented for 7 patients). Of the 115 irradiated patients, 57 were irradiated before tumor excision and 52 after tumor excision.[45]
  - In this nonrandomized comparison, the sequencing of radiation therapy before definitive resection was associated with a statistically significant improvement in local recurrence-free survival rates, compared with definitive surgery before radiation therapy.
  - Omission of radiation therapy was associated with an inferior outcome.
  - Outcomes for patients are described in Table 13.
  Table 13. Effects of Radiation Therapy Timing on Outcomes of Patients With Synovial Sarcoma
  Radiation Therapy | Patients (No.) | 5-Year EFS Rate | 5-Year OS Rate | 5-Year Local Recurrence-Free Survival Rate
  No radiation therapy | 23 | 44% | 57% | 76%
  Radiation therapy before surgery | 57 | 70% | 83% | 98%
  Radiation therapy after surgery | 52 | 73% | 82% | 86%
  EFS = event-free survival; OS = overall survival.

#### Recurrent synovial sarcoma NOS

For patients with recurrent synovial sarcoma, the survival rate after relapse is poor (30%–40% at 5 years). Factors associated with outcome after relapse include duration of first remission (> or ≤ 18 months) and lack of a second remission.[46,47]

In a German experience, surgical resection of metastatic disease was the most common way to achieve a second complete remission.[47] Maintenance chemotherapy with oral trofosfamide, idarubicin, and etoposide or oral cyclophosphamide and intravenous vinblastine was administered on an individual basis.

A consortium of six European referral centers reported a retrospective review of patients younger than 21 years with recurrent synovial sarcoma. Among 41 patients, the first relapses occurred within 3 to 132 months (median, 18 months) after first diagnoses. The relapses were local in 34% of patients, metastatic in 54%, and both in 12%. Treatments at first relapse included surgery in 56% of patients, radiation therapy in 34%, and systemic therapy in 88%. In all, 36 patients received second-line medical treatment, which included chemotherapy in 32 patients (with 10 different regimens) and targeted therapy in 4 patients. No patient was included in early-phase clinical trials as second-line therapy. The overall response rate was 42%. The median EFS was 12 months, and the postrelapse 5-year EFS rate was 15.8%. The median OS was 30 months, and the postrelapse 5-year OS rate was 22.2%. In a Cox multivariable regression analysis, OS was significantly associated with time and type of relapse.[48]

Radiation therapy (stereotactic body radiation therapy) can be used to target select pulmonary metastases. This is usually considered after a minimum of one resection to confirm metastatic disease. Radiation therapy is particularly appropriate for patients with lesions that threaten air exchange because of their location adjacent to bronchi or cause pain by invading the chest wall.[49]

Between 70% to 80% of synovial sarcomas express NY-ESO-1, an immunogenic cancer testis antigen.[50] NY-ESO-1 can be targeted with adoptive transfer of T cells engineered to express NY-ESO-1c259, an affinity-enhanced T-cell receptor (TCR) targeting NY-ESO-1/LAGE1a.[51] The procedure to produce the genetically engineered T cells restricts their reactivity to a single HLA type. All clinical trials of this technology chose HLA-A*02 as the initial target and limited eligibility to patients whose tumors expressed NY-ESO-1 and who had HLA-A*02. In a multi-institutional trial, confirmed antitumor responses occurred in 50% of patients (6 of 12) and were characterized by tumor shrinkage over several months. Circulating NY-ESO-1c259 T cells were present postinfusion in all patients, and the cells persisted for at least 6 months in all responders.[52]

An open-label, international, phase II study enrolled patients with previously treated metastatic or unresectable synovial sarcoma and myxoid round cell liposarcoma.[53] Fifty-two patients with HLA-A*02 and tumors that expressed melanoma-associated antigen A4 (MAGE-A4) received a single intravenous dose of afamitresgene autoleucel (afami-cel) after lymphodepletion. Afami-cel is a MAGE-A4–directed, genetically modified, autologous T-cell immunotherapy. The overall response rate (the primary end point of the study) was 37% (19 of 52; 95% CI, 24%–51%), 39% (17 of 44; 95% CI, 24%–55%) for patients with synovial sarcoma, and 25% (2 of 8; 95% CI, 3%–65%) for patients with myxoid round cell liposarcoma. Cytokine release syndrome and cytopenias were the most frequent side effects. The authors concluded that afami-cel treatment resulted in durable responses in heavily pretreated eligible patients with synovial sarcoma.[53] These data led to FDA approval of afami-cel in adults with unresectable or metastatic synovial sarcoma who have received prior chemotherapy, are HLA-A*02 positive, and whose tumors express the MAGE-A4 antigen.

#### Treatment options under clinical evaluation

Information about National Cancer Institute (NCI)-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

### Epithelioid Sarcoma

Epithelioid sarcoma is a rare mesenchymal tumor of uncertain histogenesis that displays multilineage differentiation.[54]

#### Clinical presentation

Epithelioid sarcoma commonly presents as a slowly growing firm nodule based in the deep soft tissue. The proximal type predominantly affects adults and involves the axial skeleton and proximal sites. The tumor is highly aggressive and has a propensity for lymph node metastases.

#### Genomic alterations

Epithelioid sarcoma is characterized by inactivation of the SMARCB1 gene, which is present in both conventional and proximal types of epithelioid sarcoma.[55] This abnormality leads to increased dependence on EZH2 and tumor formation.[56]

#### Treatment of epithelioid sarcoma

Treatment options for epithelioid sarcoma include the following:

1. Surgery with or without chemotherapy and/or radiation therapy.
2. Targeted therapy.

##### Surgery with or without chemotherapy and/or radiation therapy

Surgical removal of primary and recurrent tumor(s) is the most effective treatment.[57][Level of evidence C1] Because of the propensity of this disease to have occult metastasis to the lymph nodes, sentinel lymph node biopsy is recommended for epithelioid sarcoma of the extremities or buttocks in the absence of clinically (by imaging or physical examination) enlarged lymph nodes.[58]

Evidence (surgery with or without chemotherapy and/or radiation therapy):

1. In a German CWS retrospective analysis of 67 children, adolescents, and young adults (median age, 14 years) with epithelioid sarcoma, 53 patients presented with localized disease and 14 patients presented with metastatic disease.[59][Level of evidence C1] Fifty-eight of 67 patients were treated with primary resections. Resections were microscopically complete in 35 patients, microscopically incomplete in 12 patients, and macroscopically incomplete in 20 patients. Forty-nine patients received chemotherapy, and 33 patients received radiation therapy.
  - Complete remission was achieved in 45 of 53 patients (85%) with localized disease.
  - Twenty-seven patients with localized disease had local (n = 16), metastatic (n = 6), or combined (n = 4) relapses after a median time of 0.9 years (range, 0.1–2.3 years) after complete response of disease (45 of 63).
  - Patients with localized disease had a 5-year EFS rate of 35% (95% CI, ±12%) and an OS rate of 48% (95% CI, ±14%).
  - Patients with metastatic disease had a 5-year EFS rate of 7% (95% CI, ±14%) and an OS rate of 9% (95% CI, ±16%).
  - Smaller tumor size, lower IRS group, less tumor invasiveness, negative nodal status, and microscopically complete resection correlated with a favorable prognosis in patients with localized disease.
2. A retrospective analysis reviewed COG and EpSSG prospective clinical trials that enrolled patients younger than 30 years with epithelioid sarcoma.[60][Level of evidence B4] The analysis identified 63 patients who were treated between July 2005 and November 2015. Patients were stratified into three risk groups using a combination of clinical features and treatment received. Low-risk patients (n = 34) underwent surgery with or without radiation therapy and included predominantly patients with nonmetastatic widely or marginally resected tumors 5 cm or smaller. The intermediate-risk group included patients (n = 16) with nonmetastatic, high-grade, and larger than 5 cm tumors or unresectable tumors. Patients with nodal or distant metastatic disease were at high risk (n = 13) , regardless of tumor grade or size.
  - Partial responses were observed in 11 of 22 patients (50%) who received neoadjuvant therapy.
  - Events were local recurrence (n = 10) and distant recurrence (n = 15).
  - The estimated 5-year OS rates were 86.4% for low-risk patients, 63.5% for intermediate-risk patients, and 0% for high-risk patients.
  - Locoregional nodal involvement, invasive tumor, high grade, and lesser extent of resection predicted poorer EFS in patients without metastases.
3. A review of 30 pediatric patients with epithelioid sarcoma (median age at presentation, 12 years) reported the following results:[61]
  - Responses to chemotherapy were reported in 40% of patients using sarcoma-based treatment regimens.
  - Sixty percent of patients were alive at 5 years after initial diagnosis.
4. A single-institution retrospective review of 20 patients, which included children and adults (median age, 27.3 years), reported the following:[57]
  - There was no difference in the probability of recurrence between patients who received chemotherapy and those who did not receive chemotherapy.
  - The authors suggested that radiation therapy may be useful.

##### Targeted therapy

Evidence (tazemetostat):

1. In a phase II trial of 62 adult patients with epithelioid sarcoma and documented loss of INI1 by immunohistochemistry or biallelic SMARCB1 (the gene that encodes INI1) alterations, tazemetostat showed clinical activity.[62]
  - There were 9 of 62 confirmed partial responses, with an objective response rate of 15% and a disease control rate of 26%.

In January 2020, the U.S. Food and Drug Administration (FDA) granted accelerated approval to tazemetostat for adult and pediatric patients aged 16 years and older with metastatic or locally advanced epithelioid sarcoma who were not eligible for complete resection.

#### Treatment options under clinical evaluation for epithelioid sarcoma

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- PEPN2121 (NCT05286801) (https://www.cancer.gov/clinicaltrials/NCT05286801) (Tiragolumab and Atezolizumab for the Treatment of Relapsed or Refractory SMARCB1- or SMARCA4-Deficient Tumors): This study is evaluating the combination of a PD-L1 targeting antibody (atezolizumab) with a TIGIT targeting antibody (tiragolumab) for patients with SMARCB1- or SMARCA4-deficient tumors. Patients with epithelioid sarcoma may be eligible for this study.

### Alveolar Soft Part Sarcoma

Alveolar soft part sarcomas account for 1.4% of soft tissue sarcomas in patients younger than 20 years (see Table 1).

#### Clinical presentation

The median age at presentation is 25 years for patients with alveolar soft part sarcoma. This tumor most commonly arises in the extremities but can occur in the oral and maxillofacial region.[63-65] Alveolar soft part sarcoma in children can present with evidence of metastatic disease.[66] Delayed metastases to the brain and lung are uncommon.[63]

In a series of 61 patients with alveolar soft part sarcoma who were treated in four consecutive CWS trials and the Soft Tissue Sarcoma Registry (SoTiSaR), 46 patients presented with localized disease and 15 patients had evidence of metastasis at diagnosis.[67]

Sixty-nine patients younger than 30 years with alveolar soft part sarcoma were treated between 1980 and 2014 at four major institutions. The median age at diagnosis was 17 years, and 64% of patients were female. The most common site of disease was the lower extremity, and 26 patients had an ASPSCR1::TFE3 gene translocation.[68]

#### Genomic alterations

This tumor of uncertain histogenesis is characterized by a consistent chromosomal translocation t(X;17)(p11.2;q25) that fuses the ASPSCR1 gene with the TFE3 gene.[69,70]

#### Prognosis

Alveolar soft part sarcoma in children may have an indolent course.[66] Patients with alveolar soft part sarcoma may relapse several years after a prolonged period of apparent remission.[67,71]

- In a series of 19 treated patients with alveolar soft part sarcoma, one study reported a 5-year OS rate of 80%. The OS rate was 91% for patients with localized disease, 100% for patients with tumors 5 cm or smaller, and 31% for patients with tumors larger than 5 cm.[72]
- In another series of 33 patients, the OS rate was 68% at 5 years from diagnosis and 53% at 10 years from diagnosis. Survival was better for patients with smaller tumors (≤5 cm) and completely resected tumors.[73][Level of evidence C1]
- A retrospective review of children and young adults younger than 30 years (median age, 17 years; range, 1.5–30 years) from four institutions identified 69 patients treated primarily with surgery between 1980 and 2014.[68][Level of evidence C1] The ASPSCR1::TFE3 translocation was present in all 26 patients tested. There were 19 patients with IRS group I tumors (28%), 7 patients with IRS group II tumors (10%), 5 patients with IRS group III tumors (7%), and 38 patients with IRS group IV tumors (55%). The 5-year EFS rate was 80%, and the OS rate was 87% for the 31 patients with localized tumors (IRS postsurgical groups I, II, and III). The 5-year EFS rate was 7%, and the OS rate was 61% for the 38 patients with metastatic tumors (IRS group IV).
- In a series of patients treated on consecutive studies from Germany, 15 of 61 patients (25%) presented with metastases, often miliary in nature. Despite lack of response to chemotherapy, the 5-year OS rate was 61%, with an EFS rate of 20%.[67]

#### Treatment of alveolar soft part sarcoma

Treatment options for alveolar soft part sarcoma include the following:

1. Surgery with or without radiation therapy and chemotherapy.[29,30]
2. Targeted therapy (tyrosine kinase inhibitors and checkpoint inhibitors).[74]

##### Surgery with or without radiation therapy and chemotherapy

The standard treatment approach is complete resection of the primary lesion.[72] If complete excision is not feasible, radiation therapy is administered.

Evidence (surgery with or without chemotherapy):

1. A study from China reported on 18 patients with alveolar soft part sarcoma of the oral and maxillofacial region. Fifteen patients were younger than 30 years. Surgical removal with negative margins was the primary treatment.[65][Level of evidence C2]
  - All patients survived, and only one patient had metastatic disease recurrence.
2. In a series of patients treated on consecutive studies from Germany, the following was reported:[67]
  - Progression-free survival (PFS) for patients without metastases on presentation appeared to improve with complete resection of the primary tumor.
  - The 5-year EFS rate was 100% for patients with completely resected tumors, compared with 50% for patients with microscopic or gross residual disease.
3. In a series of 51 pediatric patients aged 0 to 21 years with alveolar soft part sarcoma, the following was reported:[63][Level of evidence C1]
  - The OS rate was 78% at 10 years, and the EFS rate was about 63%.
  - Patients with localized disease (n = 37) had a 10-year OS rate of 87%.
  - The 14 patients with metastases at diagnosis had a 10-year OS rate of 44%, partly resulting from the surgical removal of the primary tumor and lung metastases in some patients.
  - Only 3 of 18 patients (17%) with measurable disease had a response to conventional antisarcoma chemotherapy, but two of four patients treated with sunitinib had a partial response.

##### Targeted therapy

Studies of targeted therapy (tyrosine kinase inhibitors and checkpoint inhibitors) have been done.

Sunitinib

Evidence (sunitinib):

1. A small retrospective study of nine adult patients with metastatic alveolar soft part sarcoma treated with sunitinib reported partial responses in five patients and stable disease in two patients.[75][Level of evidence C3]
2. In another study, 15 adult patients with alveolar soft part sarcoma were treated with sunitinib. Five patients were treated with sunitinib for longer than 2 years.[76][Level of evidence C1]
  - Six patients experienced partial responses.
  - The median PFS was 19 months, and the median OS was 56 months.
  - The 5-year OS rate was 49%.

Cediranib

Cediranib is an inhibitor of all three known vascular epidermal growth factor receptors.

Evidence (cediranib):

1. In a pediatric phase II trial of cediranib, using 70% of the adult maximum tolerated dose in patients younger than 16 years, the following was reported:[77][Level of evidence B4]
  - Five of seven patients had stable disease for 14 months or longer.
2. An international group performed a double-blind, placebo-controlled, randomized, phase II trial of cediranib in adolescent and adult patients with alveolar soft part sarcoma.[78][Level of evidence A1]
  - Median percentage change in sum of target marker lesion diameters for the evaluable population was -8.3% (interquartile range [IQR], -26.5 to 5.9) for patients who received cediranib therapy, compared with 13.4% (IQR, 1.1–21.3) for patients who received the placebo (one-sided P = .0010).
  - The authors concluded that cediranib is an active agent in patients with alveolar soft part sarcoma.
3. In a phase II trial of cediranib, 15 of 43 adult patients (35%) with metastatic alveolar soft part sarcoma had partial responses.[79][Level of evidence C3]

Pazopanib

Evidence (pazopanib):

1. In an open-label trial that evaluated the efficacy of pazopanib in six adult patients, one patient achieved a partial response and five patients had stable disease.[80]
2. Another trial included 30 adult patients who were treated with pazopanib.[81]
  - One patient experienced a complete response, seven patients experienced partial responses, and 17 patients had stable disease.
  - The median PFS was 13.6 months.

Axitinib and pembrolizumab

Axitinib is a vascular endothelial growth factor receptor tyrosine kinase inhibitor. Pembrolizumab is an anti–PD-1 immune checkpoint inhibitor.

Evidence (axitinib and pembrolizumab):

1. In one trial, adult patients with advanced sarcomas were treated with a combination of axitinib and pembrolizumab.[74]
  - For the 12 patients with alveolar soft part sarcoma, the 3-month PFS rate was 73%.
  - Six of eleven patients with evaluable disease had partial responses to axitinib.

Atezolizumab

Atezolizumab is a monoclonal antibody directed against PD-1 and PD-L1.

Evidence (atezolizumab):

1. In a phase II trial, 52 patients older than 2 years with advanced alveolar soft part sarcoma were treated with atezolizumab.[82]
  - Nineteen patients experienced a response, 18 had partial responses and 1 had a complete response.
  - Based on these data, the FDA approved the use of atezolizumab in children older than 2 years with unresectable or metastatic alveolar soft part sarcoma.

##### Other therapies

There have been sporadic reports of objective responses to treatment with interferon-alpha and bevacizumab.[63,83,84]

Because these tumors are rare, all children with alveolar soft part sarcoma should be considered for enrollment in prospective clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

#### Treatment options under clinical evaluation for alveolar soft part sarcoma

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

### Clear Cell Sarcoma NOS

Clear cell sarcoma (formerly called malignant melanoma of soft parts) is a rare soft tissue sarcoma that typically involves the deep soft tissues of the extremities. It is also called clear cell sarcoma of tendons and aponeuroses. The tumor often affects adolescents and young adults.

#### Clinical presentation

The tumor most commonly affects the lower extremity, particularly the foot, heel, and ankle.[85,86] It has a high propensity for nodal dissemination, especially metastases to regional lymph nodes (12%–43%).[86,87]

The tumor typically has an indolent clinical course. Patients who have small, localized tumors with low mitotic rate and intermediate histological grade have the best outcomes.[88]

#### Genomic alterations

Clear cell sarcoma of soft tissue is characterized by EWSR1::ATF1 or EWSR1::CREB1 gene fusions.[89,90]

#### Treatment of clear cell sarcoma of soft tissue

Treatment options for clear cell sarcoma of soft tissue include the following:

1. Surgery with or without radiation therapy.[29,30]
2. Targeted therapy.

##### Surgery with or without radiation therapy

Surgery with or without radiation therapy is the treatment of choice and offers the best chance for cure.

Evidence (surgery with or without radiation therapy):

1. In a series of 28 pediatric patients reported by the Italian and German Soft Tissue Cooperative Studies, the median age at diagnosis was 14 years and the lower extremity was the most common primary site (50%).[91]; [92][Level of evidence C2]
  - In this series, 12 of 13 patients with completely resected tumors were cured.
  - For patients with more advanced disease, the outcome is poor and chemotherapy is rarely effective.

##### Targeted therapy

Evidence (targeted therapy):

1. In a study by the European Organization for Research and Treatment of Cancer, 26 patients with clear cell sarcoma who had metastatic disease and documented EWSR1 rearrangements were treated with crizotinib.[93]
  - One patient had a partial response, and 17 patients had stable disease.

### Extraskeletal Myxoid Chondrosarcoma

Extraskeletal myxoid chondrosarcoma is relatively rare among soft tissue sarcomas, representing only 2.3% of all soft tissue sarcomas.[94] It has been reported in children and adolescents.[95]

The tumor has traditionally been considered to have low-grade malignant potential.[96] However, reports from large institutions showed that extraskeletal myxoid chondrosarcoma has significant malignant potential, especially if patients are monitored for a long time.[97,98] Patients tend to have slow protracted courses. Nodal involvement has been well described. Local recurrence (57%) and metastatic spread to lungs (26%) have been reported.[98]

#### Genomic alterations

Extraskeletal myxoid chondrosarcoma is a multinodular neoplasm. The rounded cells are arranged in cords and strands in a chondroitin sulfate myxoid background. Several cytogenetic abnormalities have been identified (see Table 2), with the most frequent being the EWSR1::NR4A3 gene fusion.[99]

#### Treatment of extraskeletal myxoid chondrosarcoma

Treatment options for extraskeletal myxoid chondrosarcoma include the following:

1. Surgery.
2. Radiation therapy.

Aggressive local control and resection of metastases led to OS rates of 87% at 5 years and 63% at 10 years. Tumors were relatively resistant to radiation therapy.[97] The therapeutic benefit of chemotherapy has not been established.

There may be potential genetic targets for small molecules, but these need to be studied as part of a clinical trial. In an adult study, six of ten patients who received sunitinib achieved partial responses.[100]

### Extraskeletal Ewing Sarcoma

Almost one-fifth of patients with Ewing sarcoma will present with nonbone primary sites (extraosseous). Treatment for this tumor is the same as it is for patients with bone primary tumors.[101] For more information, see Ewing Sarcoma and Undifferentiated Small Round Cell Sarcomas of Bone and Soft Tissue Treatment.

### Desmoplastic Small Round Cell Tumor

Desmoplastic small round cell tumor is a rare primitive sarcoma.

#### Clinical presentation

Desmoplastic small round cell tumor most frequently involves the peritoneum in the abdomen, pelvis, and/or peritoneum into the scrotal sac, but it may occur in the kidney or other solid organs.[102-106] Dozens to hundreds of intraperitoneal implants are often found. The tumor occurs predominantly in males (85%) and may spread to the lungs and elsewhere.[106,107]

#### Diagnostic evaluation

A large single-institution series of 65 patients compared computed tomography (CT) scans (n = 54) with positron emission tomography (PET)-CT scans (n = 11). PET-CT scans produced very few false-negative results and detected metastatic sites missed on conventional CT scans.[107]

#### Genomic alterations

Cytogenetic studies of these tumors have demonstrated the recurrent translocation t(11;22)(p13;q12), which has been characterized as a fusion of the WT1 and EWSR1 genes.[105,108] The EWSR1::WT1 fusion confirms the diagnosis of desmoplastic small round cell tumor. The average tumor variant burden is low for desmoplastic small round cell tumor (<1 variant per megabase), and recurring gene alterations other than the EWSR1::WT1 fusion are uncommon.[109] A small percentage of cases (approximately 3%) have activating variants in FGFR4, with amplification of FGFR4 observed at similar frequency.[109,110] Inactivating variants in TP53 and ARID1A are observed in a small percentage of desmoplastic small round cell tumor cases.[109,110]

#### Prognosis

The overall prognosis for patients with desmoplastic small round cell tumor remains extremely poor, with reported rates of death at 90%. Greater than 90% tumor resection either at presentation or after preoperative chemotherapy may be a favorable prognostic factor for OS.[111,112]; [113][Level of evidence C1] Response to neoadjuvant chemotherapy and complete resection (near 100%) is associated with improved outcome.[106,114]

#### Treatment of desmoplastic small round cell tumor

There is no standard approach to the treatment of desmoplastic small round cell tumor.

Treatment options for desmoplastic small round cell tumor include the following:

1. Multimodality therapy (chemotherapy, surgery, and radiation therapy).
2. Surgery with hyperthermic intraperitoneal chemotherapy (HIPEC).
3. Other treatment options.

##### Multimodality therapy

Complete surgical resections are rare and usually performed in highly specialized centers, but are critical for any improved survival. Successful treatment modalities include neoadjuvant Ewing-type chemotherapy, followed by complete surgical resection of the extensive intra-abdominal tumors, followed by total abdominal radiation therapy. With this multimodality approach, survival can be achieved in 30% to 40% of patients at 5 years.[102,103,111,115-118]

##### Surgery with HIPEC

HIPEC is a local treatment method that may control more of the microscopic intra-abdominal disease. The theory is that the heated chemotherapy that is instilled in the abdominal cavity after surgical resection (at the time of surgery) provides synergistic cytotoxicity to any microscopic cells remaining in the abdomen.[119]

The addition of HIPEC to complete surgical resection (cytoreductive surgery) is a new technique first applied to children in 2006 in a phase I clinical trial. Cytoreductive surgery and HIPEC for desmoplastic small round cell tumors is part of a multidisciplinary approach and is only being done in highly specialized centers. Surgeries can last more than 12 hours, and technical aspects of this unique tumor resection should be considered.[119]

Evidence (surgery with HIPEC):

1. A single-institution phase II study showed HIPEC to be a potentially promising addition to complete surgical resection. Fourteen patients with desmoplastic small round cell tumor and five patients with other sarcomas were enrolled. These highly selected patients had tumor limited to the abdominal cavity. They demonstrated a partial response to neoadjuvant Ewing-type chemotherapy, had complete surgical resections and received HIPEC using cisplatin. They also received adjuvant total-abdominal radiation therapy followed by adjuvant chemotherapy.[119]
  - With this standardized approach, patients with desmoplastic small round cell tumors had an OS rate of 80% at 30 months and 40% at 50 months.
  - Patients with desmoplastic small round cell tumors without liver metastasis had no intra-abdominal recurrences, whereas 87% of patients with liver metastasis or portal disease had a recurrence.
2. In a retrospective study from centers in France, patients were treated with cytoreductive surgery and HIPEC. Twenty-two patients were selected, and the median age at diagnosis was 14.8 years (range, 4.2–17.6 years). Seven patients had peritoneal mesotheliomas, seven patients had desmoplastic small round cells tumors, and eight patients had other histological tumor types. A complete macroscopic resection (CC-0, where CC is completeness of cytoreduction) was achieved in 16 cases (73%). Four of the seven patients with desmoplastic small round cell tumors had complete resections.[120][Level of evidence C1]
  - Sixteen patients (72%) experienced relapses after a median time of 9.6 months (range, 1.4–86.4 months).
  - Nine patients (41%) died of relapsed disease after a median time of 5.3 months (range, 0.1–36.1 months).
3. Another study from France reviewed the use of cytoreductive surgery and HIPEC for the treatment of patients with desmoplastic small round cell tumors who had disease limited to the abdomen. In 107 patients with desmoplastic small round cell tumors, 48 had no extraperitoneal metastasis and underwent cytoreductive surgery. Of 48 patients (mean age, 22 years), 38 (79%) received preoperative and/or postoperative chemotherapy, and 23 (48%) received postoperative whole-abdominopelvic radiation therapy. Intraperitoneal chemotherapy was administered to 11 patients (23%), 2 of whom received early postoperative intraperitoneal chemotherapy (EPIC) and 9 of whom received HIPEC.[121]
  - After a median follow-up of 30 months, the median OS of the entire cohort was 42 months.
  - The 2-year OS rate was 72%, and the 5-year OS rate was 19%.
  - The 2-year disease-free survival (DFS) rate was 30%, and the 5-year DFS rate was 12%.
  - Whole-abdominopelvic radiation therapy was the only variable associated with longer peritoneal recurrence-free survival and DFS after cytoreductive surgery.
  - Of 11 patients who received intraperitoneal chemotherapy (HIPEC or EPIC), six different chemotherapy regimens were used. The survival or outcome of this group is not reported in the manuscript.
  - The influence of HIPEC/EPIC on OS and DFS was not statistically significant, but standardized regimens were not used in all patients, making results difficult to determine.
4. A single-institutional retrospective study reported on nine patients (median age, 19 years) with desmoplastic small round cell tumor. Most patients had widespread disease, including four patients with extra-abdominal disease and five patients with liver involvement. These nine patients underwent ten cytoreductive and HIPEC treatments. Additionally, seven patients also received radiation therapy, and three patients underwent stem cell transplant.[122]
  - The 3-year relapse-free survival rate was 13%, and the OS rate was 55%.
  - Therapy was often associated with prolonged hospitalizations.
  - Long-term parenteral nutrition was required in eight patients for a median of 261 days.
  - Other long-term complications included gastroparesis (n = 1), small bowel obstruction (n = 3), and hemorrhagic cystitis (n = 2).

##### Other treatment options

The Center for International Blood and Marrow Transplant Research analyzed patients with desmoplastic small round cell tumor in their registry who received consolidation with high-dose chemotherapy and autologous stem cell reconstitution.[123] While this retrospective registry analysis suggested some benefit to this approach, other investigators have abandoned the approach because of excessive toxicity and lack of efficacy.[111]

A single-institution study reported that five of five patients with recurrent desmoplastic small round cell tumor had partial responses to treatment with the combination of vinorelbine, cyclophosphamide, and temsirolimus.[124]

### Rhabdoid Tumor NOS (Extrarenal)

Malignant rhabdoid tumors were first described in children with renal tumors in 1981. These tumors were later found in a variety of extrarenal sites. These tumors are uncommon and highly malignant, especially in children younger than 2 years. For more information, see the Rhabdoid Tumors of the Kidney section in Wilms Tumor and Other Childhood Kidney Tumors Treatment.

Extrarenal (extracranial) rhabdoid tumors account for 2% of soft tissue sarcomas in patients younger than 20 years (see Table 1).

#### Genetic and genomic alterations

The first sizeable series of children with extrarenal extracranial malignant rhabdoid tumor of soft tissues came from 26 patients enrolled on the IRS I through III studies during a review of pathology material. Only five patients (19%) were alive without disease beyond 2 years.[125]

Investigation of children with atypical teratoid/rhabdoid tumors of the brain, as well as those with renal and extrarenal malignant rhabdoid tumors, found germline pathogenic variants and acquired variants of the SMARCB1 gene in all 29 tumors tested.[126] Rhabdoid tumors may be associated with germline pathogenic variants of the SMARCB1 gene and may be inherited from an apparently unaffected parent.[127] This observation was extended to 32 malignant rhabdoid tumors at all sites in patients whose mean age at diagnosis was 12 months.[128]

#### Genetic testing and surveillance

Germline analysis should be considered for individuals of all ages with rhabdoid tumors. Genetic counseling is also part of the treatment plan, given the low-but-actual risk of familial recurrence. In cases of variants, parental screening should be considered, although such screening carries a low probability of positivity. Prenatal diagnosis can be performed in situations where a specific SMARCB1 variant or deletion has been documented in the family.[127]

To date, there is little evidence regarding the effectiveness of surveillance for patients with rhabdoid tumor predisposition syndrome type 1 caused by loss-of-function germline SMARCB1 pathogenic variants. However, because of the aggressive nature of the tumors with significant lethality and young age of onset in SMARCB1 carriers with truncating variants, consensus recommendations have been developed. These recommendations were developed by a group of pediatric cancer genetic experts (including oncologists, radiologists, and geneticists). They have not been formally studied to confirm the benefit of monitoring patients with germline SMARCB1 pathogenic variants. Given the potential survival benefit of surgically resectable disease, it is postulated that early detection might improve OS.[129-131]

Surveillance for patients with germline SMARCB1 pathogenic variants includes the following:

- Brain magnetic resonance imaging (MRI) every 3 months from birth (or diagnosis) until age 5 years.
- Abdominal ultrasonography with a focus on the kidneys every 3 months.

For information about SMARCB1 and rhabdoid tumor predisposition syndrome type 1, see Rhabdoid Tumor Predisposition Syndrome Type 1.

#### Prognosis and clinical presentation

Young age and metastatic disease at presentation are associated with poor outcomes in children with extracranial rhabdoid tumors.

One study that used data from the National Cancer Database identified 202 patients (aged younger than 18 years) with non–central nervous system (CNS) malignant rhabdoid tumors. The primary site of the malignant rhabdoid tumor was soft tissue (46%), kidney (45%), and liver (9%).[132]

- The 1-year OS rate was 48.8%, and the 5-year OS rate was 35.9%.
- The multivariate analysis demonstrated that age younger than 1 year and presence of metastasis were negative prognostic indications (P = .058).
- In the cohort of surgical patients (n = 143), there was a trend for an association between the presence of residual disease and a clinically significant worse outcome (HR, 1.54; 95% CI, 0.88–2.69; P = .13).

A SEER study examined 229 patients with renal, CNS, and extrarenal malignant rhabdoid tumor. Patients aged 2 to 18 years, patients with a limited extent of tumor, and patients who received radiation therapy had favorable outcomes compared with other patients (P < .002 for each comparison). Site of the primary tumor was not prognostically significant. The OS rate was 33% at 5 years.[133]

A European registry for extracranial rhabdoid tumors identified 100 patients from 14 countries between 2009 and 2018.[134] Half of the patients were younger than 1 year at diagnosis. In 30 patients (30%), the tumor was located in the kidneys. Extracranial, extrarenal malignant rhabdoid tumor was found in 70% of patients (70 of 100), and the most common locations were in the cervical region, thoracic region, and liver. Nine patients demonstrated synchronous tumors. Distant metastases at diagnosis were present in 35% of patients (35 of 100). SMARCB1 germline pathogenic variants were detected in 21% of patients (17 of 81 evaluable). The 5-year OS rate was 45.8% (± 5.4%), and the EFS rate was 35.2% (± 5.1%). In an adjusted multivariate model, presence of a germline pathogenic variant, metastasis, and lack of a gross-total resection were the strongest significant negative predictors of outcome.

#### Treatment of extrarenal (extracranial) rhabdoid tumor

Treatment options for extrarenal (extracranial) rhabdoid tumor include the following:[135-137][Level of evidence C1]

1. Surgical removal when possible.
2. Chemotherapy as used for soft tissue sarcomas (but no single regimen is currently accepted as best).
3. Radiation therapy.

Responses to alisertib have been documented in four patients with CNS atypical teratoid/rhabdoid tumors.[138] For more information about CNS atypical teratoid/rhabdoid tumors, see Childhood Central Nervous System Atypical Teratoid/Rhabdoid Tumor Treatment.

#### Treatment options under clinical evaluation

Information about NCI-supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- PEPN2121 (NCT05286801) (https://www.cancer.gov/clinicaltrials/NCT05286801) (Tiragolumab and Atezolizumab for the Treatment of Relapsed or Refractory SMARCB1- or SMARCA4-Deficient Tumors): This study is evaluating the combination of a PD-L1 targeting antibody (atezolizumab) with a TIGIT targeting antibody (tiragolumab) for patients with SMARCB1- or SMARCA4-deficient tumors. Patients with extrarenal (extracranial) rhabdoid tumors may be eligible for this study.

### PEComa, Malignant

#### Clinical presentation

PEComas occur in various rare gastrointestinal, pulmonary, gynecological, and genitourinary sites. Soft tissue, visceral, and gynecological PEComas are more commonly seen in middle-aged female patients and are usually not associated with the tuberous sclerosis complex.[139] The disease course may be indolent.

#### Risk factors and molecular features

Benign PEComas are common in patients with tuberous sclerosis, an autosomal dominant syndrome that also predisposes to renal cell cancer and brain tumors. Tuberous sclerosis is caused by germline pathogenic inactivation of either TSC1 (9q34) or TSC2 (16p13.3), and the same tumor suppressor genes are inactivated somatically in sporadic PEComas.[140] Inactivation of either gene results in stimulation of the mTOR pathway, providing the basis for the treatment of nonsurgically curable tumors with similar genetic inactivation (lymphangioleiomyomatosis and angiomyolipoma) with mTOR inhibitors.[141,142] A small proportion of PEComas have TFE3 rearrangements with fusions involving various genes, including SFPQ and RAD51B.[143]

#### Prognosis

Most PEComas have a benign clinical course, but malignant behavior has been reported and can be predicted based on the size of the tumor, mitotic rate, and presence of necrosis.[144]

#### Treatment of PEComas

There are no standard treatment options. Treatment may include surgery or observation followed by surgery when the tumor is large.[145]

In tumors with evidence of mTORC1 activation and TSC1 or TSC2 loss, including lymphangioleiomyomatosis and angiomyolipoma,[141] clinical activity using mTOR inhibitors, such as sirolimus, has been well documented. In a small case series, three adult patients with PEComas responded to sirolimus.[146]

In a phase II trial, 34 patients with metastatic or locally advanced malignant PEComas were treated with sirolimus protein-bound particles for injectable suspension (albumin-bound) (nab-sirolimus). Of the 31 patients eligible for efficacy analysis, 12 (39%) had a response (1 complete response and 11 partial responses), 16 (52%) had stable disease, and 3 (10%) had progressive disease. Responses were rapid and durable. The median duration of response was not reached after a median follow-up of 2.5 years. Treatment was ongoing for 7 of 12 patients who responded to treatment (range, 5.6 months to longer than 47.2 months). Tumor variant profiling was completed for 25 specimens. Eight of nine patients with TSC2 variants responded to treatment, while only 2 of 16 patients without TSC2 variants responded. In addition, responses were noted in 10 of 17 patients with phospho-S6 (pS6) expression. No response was noted in eight patients without pS6 expression. The absence of pS6 expression reflects the lack of mTORC1 activation.[147][Level of evidence C1] In 2021, the FDA approved nab-sirolimus for adult patients with PEComas.

### Undifferentiated Sarcoma

From 1972 to 2006, patients with undifferentiated soft tissue sarcoma were eligible for participation in rhabdomyosarcoma trials coordinated by the IRS group and the COG. The rationale was that patients with undifferentiated soft tissue sarcoma had sites of disease and outcomes that were similar to those in patients with alveolar rhabdomyosarcoma. Therapeutic trials for adults with soft tissue sarcoma include patients with undifferentiated soft tissue sarcoma and other histologies, which are treated similarly, using ifosfamide and doxorubicin, and sometimes with other chemotherapy agents, surgery, and radiation therapy.

In the COG ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) trial, patients with high-grade undifferentiated sarcoma were treated with an ifosfamide- and doxorubicin-based regimen. Results for the patients with high-grade undifferentiated sarcoma were reported together with all high-grade soft tissue sarcomas in the trial. The estimated 5-year EFS rate was 64% and the OS rate was 77% for sarcomas classified as high grade by the Fédération Nationale des Centres de Lutte Contre Le Cancer (FNCLC).[5][Level of evidence C1]

In a report of 32 patients with undifferentiated soft tissue sarcomas who were enrolled on the ARST0332 (NCT00346164) (https://www.cancer.gov/clinicaltrials/NCT00346164) trial, the median age at enrollment was 13.6 years, and two-thirds of the patients were male. The most common primary sites were the paraspinal region and extremities. Five patients presented with metastatic disease.[148]

- The 5-year EFS rate was 71%, and the OS rate was 83%.
- Of the nine children with low-risk disease (localized low-grade resected disease or localized high-grade disease <5 cm resected with negative margins) who were treated with surgery or radiation therapy only, the 5-year EFS rate was 65% and the OS rate was 100%, suggesting that patients with low-risk disease can be salvaged if the disease recurs.
- The remaining 23 patients had either intermediate-risk disease (resected high-grade tumor >5 cm, unresected high-grade tumor >5 cm) or high-risk disease (metastasis to lymph nodes or distant sites) and were treated with chemoradiation therapy and delayed surgery when feasible. The 5-year EFS rate was 73%, and the OS estimate was 77%.
- Copy number aberrations were common, most frequently involving loss of 1p (25%), gain of 1q (25%), gain of chromosome 8 (25%), and gain of chromosome 2 (16%). These alterations were more commonly seen in patients with intermediate-risk or high-risk tumors, and there was a strong association between loss of chromosome 1p or gain of chromosome 1q and inferior clinical outcomes. Co-occurrence of 1q gain and 1p loss was associated with a particularly poor clinical outcome (5-year EFS and OS rates of 20%). Next-generation sequencing identified oncogenic fusions in eight of ten tumor samples, which included BCOR and CIC rearrangements, as well as COL1A1::PDGFB, KIAA1549::BRAF, and SAMD5::SASH1 gene fusions.

### Pleomorphic Sarcoma, Undifferentiated (Malignant Fibrous Histiocytoma)

At one time, malignant fibrous histiocytoma was the single most common histotype among adults with soft tissue sarcomas. Since it was first recognized in the early 1960s, malignant fibrous histiocytoma has been controversial, in terms of both its histogenesis and its validity as a clinico-pathological entity. The World Health Organization (WHO) classification no longer includes malignant fibrous histiocytoma as a distinct diagnostic category but rather as a subtype of an undifferentiated pleomorphic sarcoma.[149,150]

This entity accounts for 2% to 6% of all childhood soft tissue sarcomas.[151]

#### Clinical presentation

These tumors occur mainly in the second decade of life. In a series of ten patients, the median age was 10 years, and the tumor was most commonly located in the extremities. In this series, all tumors were localized, and five of nine patients (for whom follow-up was available) were alive and in first remission.[151]

In another series of 17 pediatric patients with malignant fibrous histiocytoma (now classified as undifferentiated pleomorphic sarcoma), the median age at diagnosis was 5 years and the extremities were involved in eight cases.[152] All patients with metastatic disease died, and two patients experienced a clinical response to a doxorubicin-based regimen.

For more information about the treatment of malignant fibrous histiocytoma of bone, see Osteosarcoma and Undifferentiated Pleomorphic Sarcoma of Bone Treatment.

#### Risk factors

These tumors can arise in previously irradiated sites or as a second malignancy in patients with retinoblastoma.[153]

#### Molecular features

An analysis of 70 patients who were diagnosed with malignant fibrous histiocytosis of no specific type, storiform or pleomorphic malignant fibrous histiocytoma, pleomorphic sarcoma, or undifferentiated pleomorphic sarcoma showed a highly complex karyotype with no specific recurrent aberrations.[154]

Undifferentiated sarcomas with 12q13–15 amplification, including MDM2 and CDK4, are best classified as dedifferentiated liposarcomas.[154] The relationship between this tumor and the family of undifferentiated/unclassified tumors with spindle cell morphology remains relatively undefined.

#### Treatment of newly diagnosed pleomorphic sarcoma

For information about the treatment of undifferentiated pleomorphic sarcoma of bone, see Osteosarcoma and Undifferentiated Pleomorphic Sarcoma of Bone Treatment.

#### Treatment of recurrent or refractory pleomorphic sarcoma

Treatment options for recurrent or refractory pleomorphic sarcoma include the following:

1. Pembrolizumab.

The Sarcoma Alliance for Research through Collaboration conducted a phase II trial of the checkpoint inhibitor pembrolizumab in patients aged 18 years and older with recurrent soft tissue sarcoma.[155][Level of evidence C3]

- Seven of 40 patients (18%) with soft tissue sarcoma had an objective response.
- Four of ten patients (40%) with undifferentiated pleomorphic sarcoma, two of ten patients (20%) with liposarcoma, and one of ten patients (10%) with synovial sarcoma had objective responses.
- No patients with leiomyosarcoma (n = 10) had an objective response.

### Intracranial Mesenchymal Tumor

Intracranial mesenchymal tumor, with the FET::CREB gene fusion, has previously been called angiomatoid fibrous histiocytoma (AFP) or intracranial myxoid mesenchymal tumor. The molecular findings suggest that these tumors are histological variants of intracranial mesenchymal tumor.[156] In one study, the tumors of 20 patients were separated into two epigenetic subgroups. Group A tumors clustered nearest to but independent of solitary fibrous tumor and occurred in adolescents and young adults. Group B tumors clustered nearest to but independent of clear cell sarcoma and occurred in children. Patients with group B tumors had an inferior survival compared with patients with group A tumors (4.5 vs. 49 months; P = .001).[157]

### Round Cell Sarcoma, Undifferentiated

#### Undifferentiated small round cell sarcomas with BCOR genetic alterations

See the sections on Undifferentiated Small Round Cell Sarcomas With BCOR Genetic Alterations and Genomics of Ewing Sarcoma in Ewing Sarcoma and Undifferentiated Small Round Cell Sarcomas of Bone and Soft Tissue Treatment.

#### Undifferentiated small round cell sarcomas with CIC genetic alterations

See the sections on Undifferentiated Small Round Cell Sarcomas With CIC Genetic Alterations and Genomics of Ewing Sarcoma in Ewing Sarcoma and Undifferentiated Small Round Cell Sarcomas of Bone and Soft Tissue Treatment.

#### Undifferentiated small round cell sarcomas with EWSR1::non-ETS fusions

See the Undifferentiated Small Round Cell Sarcomas With EWSR1::non-ETS Fusions section in Ewing Sarcoma and Undifferentiated Small Round Cell Sarcomas of Bone and Soft Tissue Treatment.

### References

Wilkes D, Charitakis K, Basson CT: Inherited disposition to cardiac myxoma development. Nat Rev Cancer 6 (2): 157-65, 2006.16491075
Carney JA, Young WF: Primary pigmented nodular adrenocortical disease and its associated conditions. Endocrinologist 2: 6-21, 1992.
Ryan MW, Cunningham S, Xiao SY: Maxillary sinus melanoma as the presenting feature of Carney complex. Int J Pediatr Otorhinolaryngol 72 (3): 405-8, 2008.18082273
Sultan I, Rodriguez-Galindo C, Saab R, et al.: Comparing children and adults with synovial sarcoma in the Surveillance, Epidemiology, and End Results program, 1983 to 2005: an analysis of 1268 patients. Cancer 115 (15): 3537-47, 2009.19514087
Spunt SL, Million L, Chi YY, et al.: A risk-based treatment strategy for non-rhabdomyosarcoma soft-tissue sarcomas in patients younger than 30 years (ARST0332): a Children's Oncology Group prospective study. Lancet Oncol 21 (1): 145-161, 2020.31786124
Wang JG, Li NN: Primary cardiac synovial sarcoma. Ann Thorac Surg 95 (6): 2202-9, 2013.23647858
Chirmade PC, Parikh S, Anand A, et al.: Primary pleuropulmonary synovial sarcoma with brain metastases in a paediatric patient: an unusual presentation. Adv Respir Med 85 (4): 206-210, 2017.28871588
Frazier AA, Franks TJ, Pugatch RD, et al.: From the archives of the AFIP: Pleuropulmonary synovial sarcoma. Radiographics 26 (3): 923-40, 2006 May-Jun.16702463
Essary LR, Vargas SO, Fletcher CD: Primary pleuropulmonary synovial sarcoma: reappraisal of a recently described anatomic subset. Cancer 94 (2): 459-69, 2002.11905413
Pappo AS, Fontanesi J, Luo X, et al.: Synovial sarcoma in children and adolescents: the St Jude Children's Research Hospital experience. J Clin Oncol 12 (11): 2360-6, 1994.7964951 95054260
Ferrari A, De Salvo GL, Oberlin O, et al.: Synovial sarcoma in children and adolescents: a critical reappraisal of staging investigations in relation to the rate of metastatic involvement at diagnosis. Eur J Cancer 48 (9): 1370-5, 2012.22322070
Scheer M, Blank B, Bauer S, et al.: Synovial sarcoma disease characteristics and primary tumor sites differ between patient age groups: a report of the Cooperative Weichteilsarkom Studiengruppe (CWS). J Cancer Res Clin Oncol 146 (4): 953-960, 2020.31932909
van de Rijn M, Barr FG, Collins MH, et al.: Absence of SYT-SSX fusion products in soft tissue tumors other than synovial sarcoma. Am J Clin Pathol 112 (1): 43-9, 1999.10396284 99324606
Krsková L, Sumerauer D, Stejskalová E, et al.: A novel variant of SYT-SSX1 fusion gene in a case of spindle cell synovial sarcoma. Diagn Mol Pathol 16 (3): 179-83, 2007.17721327
Su L, Sampaio AV, Jones KB, et al.: Deconstruction of the SS18-SSX fusion oncoprotein complex: insights into disease etiology and therapeutics. Cancer Cell 21 (3): 333-47, 2012.22439931
Arnold MA, Arnold CA, Li G, et al.: A unique pattern of INI1 immunohistochemistry distinguishes synovial sarcoma from its histologic mimics. Hum Pathol 44 (5): 881-7, 2013.23245672
Vlenterie M, Ho VK, Kaal SE, et al.: Age as an independent prognostic factor for survival of localised synovial sarcoma patients. Br J Cancer 113 (11): 1602-6, 2015.26554650
Smolle MA, Parry M, Jeys L, et al.: Synovial sarcoma: Do children do better? Eur J Surg Oncol 45 (2): 254-260, 2019.30077520
Okcu MF, Munsell M, Treuner J, et al.: Synovial sarcoma of childhood and adolescence: a multicenter, multivariate analysis of outcome. J Clin Oncol 21 (8): 1602-11, 2003.12697886
Brecht IB, Ferrari A, Int-Veen C, et al.: Grossly-resected synovial sarcoma treated by the German and Italian Pediatric Soft Tissue Sarcoma Cooperative Groups: discussion on the role of adjuvant therapies. Pediatr Blood Cancer 46 (1): 11-7, 2006.16292743
Stanelle EJ, Christison-Lagay ER, Healey JH, et al.: Pediatric and adolescent synovial sarcoma: multivariate analysis of prognostic factors and survival outcomes. Ann Surg Oncol 20 (1): 73-9, 2013.22878620
Lagarde P, Przybyl J, Brulard C, et al.: Chromosome instability accounts for reverse metastatic outcomes of pediatric and adult synovial sarcomas. J Clin Oncol 31 (5): 608-15, 2013.23319690
Stegmaier S, Leuschner I, Poremba C, et al.: The prognostic impact of SYT-SSX fusion type and histological grade in pediatric patients with synovial sarcoma treated according to the CWS (Cooperative Weichteilsarkom Studie) trials. Pediatr Blood Cancer 64 (1): 89-95, 2017.27621063
Scheer M, Dantonello T, Hallmen E, et al.: Primary Metastatic Synovial Sarcoma: Experience of the CWS Study Group. Pediatr Blood Cancer 63 (7): 1198-206, 2016.27003095
Orbach D, Mosseri V, Pissaloux D, et al.: Genomic complexity in pediatric synovial sarcomas (Synobio study): the European pediatric soft tissue sarcoma group (EpSSG) experience. Cancer Med 7 (4): 1384-1393, 2018.29533008
Trassard M, Le Doussal V, Hacène K, et al.: Prognostic factors in localized primary synovial sarcoma: a multicenter study of 128 adult patients. J Clin Oncol 19 (2): 525-34, 2001.11208847 21126188
Guillou L, Benhattar J, Bonichon F, et al.: Histologic grade, but not SYT-SSX fusion type, is an important prognostic factor in patients with synovial sarcoma: a multicenter, retrospective analysis. J Clin Oncol 22 (20): 4040-50, 2004.15364967
Ferrari A, Gronchi A, Casanova M, et al.: Synovial sarcoma: a retrospective analysis of 271 patients of all ages treated at a single institution. Cancer 101 (3): 627-34, 2004.15274077
Bahig H, Roberge D, Bosch W, et al.: Agreement among RTOG sarcoma radiation oncologists in contouring suspicious peritumoral edema for preoperative radiation therapy of soft tissue sarcoma of the extremity. Int J Radiat Oncol Biol Phys 86 (2): 298-303, 2013.23474110
Baldini EH, Wang D, Haas RL, et al.: Treatment Guidelines for Preoperative Radiation Therapy for Retroperitoneal Sarcoma: Preliminary Consensus of an International Expert Panel. Int J Radiat Oncol Biol Phys 92 (3): 602-12, 2015.26068493
Ferrari A, Chi YY, De Salvo GL, et al.: Surgery alone is sufficient therapy for children and adolescents with low-risk synovial sarcoma: A joint analysis from the European paediatric soft tissue sarcoma Study Group and the Children's Oncology Group. Eur J Cancer 78: 1-6, 2017.28391003
McGrory JE, Pritchard DJ, Arndt CA, et al.: Nonrhabdomyosarcoma soft tissue sarcomas in children. The Mayo Clinic experience. Clin Orthop (374): 247-58, 2000.10818984
Van Glabbeke M, van Oosterom AT, Oosterhuis JW, et al.: Prognostic factors for the outcome of chemotherapy in advanced soft tissue sarcoma: an analysis of 2,185 patients treated with anthracycline-containing first-line regimens--a European Organization for Research and Treatment of Cancer Soft Tissue and Bone Sarcoma Group Study. J Clin Oncol 17 (1): 150-7, 1999.10458228 99385410
Koscielniak E, Harms D, Henze G, et al.: Results of treatment for soft tissue sarcoma in childhood and adolescence: a final report of the German Cooperative Soft Tissue Sarcoma Study CWS-86. J Clin Oncol 17 (12): 3706-19, 1999.10577842 20044852
Pappo AS, Devidas M, Jenkins J, et al.: Phase II trial of neoadjuvant vincristine, ifosfamide, and doxorubicin with granulocyte colony-stimulating factor support in children and adolescents with advanced-stage nonrhabdomyosarcomatous soft tissue sarcomas: a Pediatric Oncology Group Study. J Clin Oncol 23 (18): 4031-8, 2005.15767644
Cecchetto G, Alaggio R, Dall'Igna P, et al.: Localized unresectable non-rhabdo soft tissue sarcomas of the extremities in pediatric age: results from the Italian studies. Cancer 104 (9): 2006-12, 2005.16161038
Pappo AS, Rao BN, Jenkins JJ, et al.: Metastatic nonrhabdomyosarcomatous soft-tissue sarcomas in children and adolescents: the St. Jude Children's Research Hospital experience. Med Pediatr Oncol 33 (2): 76-82, 1999.10398180 99326940
Brennan B, Stevens M, Kelsey A, et al.: Synovial sarcoma in childhood and adolescence: a retrospective series of 77 patients registered by the Children's Cancer and Leukaemia Group between 1991 and 2006. Pediatr Blood Cancer 55 (1): 85-90, 2010.20213848
Ferrari A, Miceli R, Rey A, et al.: Non-metastatic unresected paediatric non-rhabdomyosarcoma soft tissue sarcomas: results of a pooled analysis from United States and European groups. Eur J Cancer 47 (5): 724-31, 2011.21145727
Raney RB: Synovial sarcoma in young people: background, prognostic factors, and therapeutic questions. J Pediatr Hematol Oncol 27 (4): 207-11, 2005.15838392
Orbach D, Mc Dowell H, Rey A, et al.: Sparing strategy does not compromise prognosis in pediatric localized synovial sarcoma: experience of the International Society of Pediatric Oncology, Malignant Mesenchymal Tumors (SIOP-MMT) Working Group. Pediatr Blood Cancer 57 (7): 1130-6, 2011.21495161
Ladenstein R, Treuner J, Koscielniak E, et al.: Synovial sarcoma of childhood and adolescence. Report of the German CWS-81 study. Cancer 71 (11): 3647-55, 1993.8387883 93258746
Venkatramani R, Xue W, Randall RL, et al.: Synovial Sarcoma in Children, Adolescents, and Young Adults: A Report From the Children's Oncology Group ARST0332 Study. J Clin Oncol 39 (35): 3927-3937, 2021.34623899
Ferrari A, De Salvo GL, Brennan B, et al.: Synovial sarcoma in children and adolescents: the European Pediatric Soft Tissue Sarcoma Study Group prospective trial (EpSSG NRSTS 2005). Ann Oncol 26 (3): 567-72, 2015.25488687
Scheer M, Hallmen E, Vokuhl C, et al.: Pre-operative radiotherapy is associated with superior local relapse-free survival in advanced synovial sarcoma. J Cancer Res Clin Oncol 149 (5): 1717-1731, 2023.35687182
Ferrari A, De Salvo GL, Dall'Igna P, et al.: Salvage rates and prognostic factors after relapse in children and adolescents with initially localised synovial sarcoma. Eur J Cancer 48 (18): 3448-55, 2012.22835783
Scheer M, Dantonello T, Hallmen E, et al.: Synovial Sarcoma Recurrence in Children and Young Adults. Ann Surg Oncol 23 (Suppl 5): 618-626, 2016.27638676
Ferrari A, Orbach D, Bergamaschi L, et al.: Treatment at relapse for synovial sarcoma of children and adolescents: A multi-institutional European retrospective analysis. Pediatr Blood Cancer 71 (7): e31038, 2024.38679840
Dhakal S, Corbin KS, Milano MT, et al.: Stereotactic body radiotherapy for pulmonary metastases from soft-tissue sarcomas: excellent local lesion control and improved patient survival. Int J Radiat Oncol Biol Phys 82 (2): 940-5, 2012.21277105
Lai JP, Robbins PF, Raffeld M, et al.: NY-ESO-1 expression in synovial sarcoma and other mesenchymal tumors: significance for NY-ESO-1-based targeted therapy and differential diagnosis. Mod Pathol 25 (6): 854-8, 2012.22388761
Robbins PF, Kassim SH, Tran TL, et al.: A pilot trial using lymphocytes genetically engineered with an NY-ESO-1-reactive T-cell receptor: long-term follow-up and correlates with response. Clin Cancer Res 21 (5): 1019-27, 2015.25538264
D'Angelo SP, Melchiori L, Merchant MS, et al.: Antitumor Activity Associated with Prolonged Persistence of Adoptively Transferred NY-ESO-1 c259T Cells in Synovial Sarcoma. Cancer Discov 8 (8): 944-957, 2018.29891538
D'Angelo SP, Araujo DM, Abdul Razak AR, et al.: Afamitresgene autoleucel for advanced synovial sarcoma and myxoid round cell liposarcoma (SPEARHEAD-1): an international, open-label, phase 2 trial. Lancet 403 (10435): 1460-1471, 2024.38554725
Chbani L, Guillou L, Terrier P, et al.: Epithelioid sarcoma: a clinicopathologic and immunohistochemical analysis of 106 cases from the French sarcoma group. Am J Clin Pathol 131 (2): 222-7, 2009.19141382
Hornick JL, Dal Cin P, Fletcher CD: Loss of INI1 expression is characteristic of both conventional and proximal-type epithelioid sarcoma. Am J Surg Pathol 33 (4): 542-50, 2009.19033866
Knutson SK, Warholic NM, Wigle TJ, et al.: Durable tumor regression in genetically altered malignant rhabdoid tumors by inhibition of methyltransferase EZH2. Proc Natl Acad Sci U S A 110 (19): 7922-7, 2013.23620515
Guzzetta AA, Montgomery EA, Lyu H, et al.: Epithelioid sarcoma: one institution's experience with a rare sarcoma. J Surg Res 177 (1): 116-22, 2012.22575361
Hawkins DS, Spunt SL, Skapek SX, et al.: Children's Oncology Group's 2013 blueprint for research: Soft tissue sarcomas. Pediatr Blood Cancer 60 (6): 1001-8, 2013.23255356
Sparber-Sauer M, Koscielniak E, Vokuhl C, et al.: Epithelioid sarcoma in children, adolescents, and young adults: Localized, primary metastatic and relapsed disease. Treatment results of five Cooperative Weichteilsarkom Studiengruppe (CWS) trials and one registry. Pediatr Blood Cancer 66 (9): e27879, 2019.31215116
Spunt SL, Francotte N, De Salvo GL, et al.: Clinical features and outcomes of young patients with epithelioid sarcoma: an analysis from the Children's Oncology Group and the European paediatric soft tissue Sarcoma Study Group prospective clinical trials. Eur J Cancer 112: 98-106, 2019.30954717
Casanova M, Ferrari A, Collini P, et al.: Epithelioid sarcoma in children and adolescents: a report from the Italian Soft Tissue Sarcoma Committee. Cancer 106 (3): 708-17, 2006.16353216
Gounder M, Schöffski P, Jones RL, et al.: Tazemetostat in advanced epithelioid sarcoma with loss of INI1/SMARCB1: an international, open-label, phase 2 basket study. Lancet Oncol 21 (11): 1423-1432, 2020.33035459
Orbach D, Brennan B, Casanova M, et al.: Paediatric and adolescent alveolar soft part sarcoma: A joint series from European cooperative groups. Pediatr Blood Cancer 60 (11): 1826-32, 2013.23857870
Ferrari A, Sultan I, Huang TT, et al.: Soft tissue sarcoma across the age spectrum: a population-based study from the Surveillance Epidemiology and End Results database. Pediatr Blood Cancer 57 (6): 943-9, 2011.21793180
Wang HW, Qin XJ, Yang WJ, et al.: Alveolar soft part sarcoma of the oral and maxillofacial region: clinical analysis in a series of 18 patients. Oral Surg Oral Med Oral Pathol Oral Radiol 119 (4): 396-401, 2015.25660276
Kayton ML, Meyers P, Wexler LH, et al.: Clinical presentation, treatment, and outcome of alveolar soft part sarcoma in children, adolescents, and young adults. J Pediatr Surg 41 (1): 187-93, 2006.16410131
Sparber-Sauer M, Seitz G, von Kalle T, et al.: Alveolar soft-part sarcoma: Primary metastatic disease and metastatic relapse occurring during long-term follow-up: Treatment results of four Cooperative Weichteilsarkom Studiengruppe (CWS) trials and one registry. Pediatr Blood Cancer 65 (12): e27405, 2018.30124238
Flores RJ, Harrison DJ, Federman NC, et al.: Alveolar soft part sarcoma in children and young adults: A report of 69 cases. Pediatr Blood Cancer 65 (5): e26953, 2018.29350467
Ladanyi M, Lui MY, Antonescu CR, et al.: The der(17)t(X;17)(p11;q25) of human alveolar soft part sarcoma fuses the TFE3 transcription factor gene to ASPL, a novel gene at 17q25. Oncogene 20 (1): 48-57, 2001.11244503 21140288
Williams A, Bartle G, Sumathi VP, et al.: Detection of ASPL/TFE3 fusion transcripts and the TFE3 antigen in formalin-fixed, paraffin-embedded tissue in a series of 18 cases of alveolar soft part sarcoma: useful diagnostic tools in cases with unusual histological features. Virchows Arch 458 (3): 291-300, 2011.21279521
Lieberman PH, Brennan MF, Kimmel M, et al.: Alveolar soft-part sarcoma. A clinico-pathologic study of half a century. Cancer 63 (1): 1-13, 1989.2642727 89089484
Casanova M, Ferrari A, Bisogno G, et al.: Alveolar soft part sarcoma in children and adolescents: A report from the Soft-Tissue Sarcoma Italian Cooperative Group. Ann Oncol 11 (11): 1445-9, 2000.11142485 21022094
Pennacchioli E, Fiore M, Collini P, et al.: Alveolar soft part sarcoma: clinical presentation, treatment, and outcome in a series of 33 patients at a single institution. Ann Surg Oncol 17 (12): 3229-33, 2010.20593242
Wilky BA, Trucco MM, Subhawong TK, et al.: Axitinib plus pembrolizumab in patients with advanced sarcomas including alveolar soft-part sarcoma: a single-centre, single-arm, phase 2 trial. Lancet Oncol 20 (6): 837-848, 2019.31078463
Stacchiotti S, Negri T, Zaffaroni N, et al.: Sunitinib in advanced alveolar soft part sarcoma: evidence of a direct antitumor effect. Ann Oncol 22 (7): 1682-90, 2011.21242589
Jagodzińska-Mucha P, Świtaj T, Kozak K, et al.: Long-term results of therapy with sunitinib in metastatic alveolar soft part sarcoma. Tumori 103 (3): 231-235, 2017.28291905
Cohen JW, Widemann BC, Derdak J, et al.: Cediranib phase-II study in children with metastatic alveolar soft-part sarcoma (ASPS). Pediatr Blood Cancer 66 (12): e27987, 2019.31502400
Judson I, Morden JP, Kilburn L, et al.: Cediranib in patients with alveolar soft-part sarcoma (CASPS): a double-blind, placebo-controlled, randomised, phase 2 trial. Lancet Oncol 20 (7): 1023-1034, 2019.31160249
Kummar S, Allen D, Monks A, et al.: Cediranib for metastatic alveolar soft part sarcoma. J Clin Oncol 31 (18): 2296-302, 2013.23630200
Kim M, Kim TM, Keam B, et al.: A Phase II Trial of Pazopanib in Patients with Metastatic Alveolar Soft Part Sarcoma. Oncologist 24 (1): 20-e29, 2019.30254189
Stacchiotti S, Mir O, Le Cesne A, et al.: Activity of Pazopanib and Trabectedin in Advanced Alveolar Soft Part Sarcoma. Oncologist 23 (1): 62-70, 2018.28754721
Chen AP, Sharon E, O'Sullivan-Coyne G, et al.: Atezolizumab for Advanced Alveolar Soft Part Sarcoma. N Engl J Med 389 (10): 911-921, 2023.37672694
Roozendaal KJ, de Valk B, ten Velden JJ, et al.: Alveolar soft-part sarcoma responding to interferon alpha-2b. Br J Cancer 89 (2): 243-5, 2003.12865909
Conde N, Cruz O, Albert A, et al.: Antiangiogenic treatment as a pre-operative management of alveolar soft-part sarcoma. Pediatr Blood Cancer 57 (6): 1071-3, 2011.21744483
Meis-Kindblom JM: Clear cell sarcoma of tendons and aponeuroses: a historical perspective and tribute to the man behind the entity. Adv Anat Pathol 13 (6): 286-92, 2006.17075294
Dim DC, Cooley LD, Miranda RN: Clear cell sarcoma of tendons and aponeuroses: a review. Arch Pathol Lab Med 131 (1): 152-6, 2007.17227118
Blazer DG, Lazar AJ, Xing Y, et al.: Clinical outcomes of molecularly confirmed clear cell sarcoma from a single institution and in comparison with data from the Surveillance, Epidemiology, and End Results registry. Cancer 115 (13): 2971-9, 2009.19402173
Coindre JM, Hostein I, Terrier P, et al.: Diagnosis of clear cell sarcoma by real-time reverse transcriptase-polymerase chain reaction analysis of paraffin embedded tissues: clinicopathologic and molecular analysis of 44 patients from the French sarcoma group. Cancer 107 (5): 1055-64, 2006.16878328
Fujimura Y, Siddique H, Lee L, et al.: EWS-ATF-1 chimeric protein in soft tissue clear cell sarcoma associates with CREB-binding protein and interferes with p53-mediated trans-activation function. Oncogene 20 (46): 6653-9, 2001.11709699
Hisaoka M, Ishida T, Kuo TT, et al.: Clear cell sarcoma of soft tissue: a clinicopathologic, immunohistochemical, and molecular analysis of 33 cases. Am J Surg Pathol 32 (3): 452-60, 2008.18300804
Ferrari A, Casanova M, Bisogno G, et al.: Clear cell sarcoma of tendons and aponeuroses in pediatric patients: a report from the Italian and German Soft Tissue Sarcoma Cooperative Group. Cancer 94 (12): 3269-76, 2002.12115360 22109434
Karita M, Tsuchiya H, Yamamoto N, et al.: Caffeine-potentiated chemotherapy for clear cell sarcoma: a report of five cases. Int J Clin Oncol 18 (1): 33-7, 2013.22041928
Schöffski P, Wozniak A, Stacchiotti S, et al.: Activity and safety of crizotinib in patients with advanced clear-cell sarcoma with MET alterations: European Organization for Research and Treatment of Cancer phase II trial 90101 'CREATE'. Ann Oncol 28 (12): 3000-3008, 2017.28950372
Tsuneyoshi M, Enjoji M, Iwasaki H, et al.: Extraskeletal myxoid chondrosarcoma--a clinicopathologic and electron microscopic study. Acta Pathol Jpn 31 (3): 439-47, 1981.7270148
Hachitanda Y, Tsuneyoshi M, Daimaru Y, et al.: Extraskeletal myxoid chondrosarcoma in young children. Cancer 61 (12): 2521-6, 1988.2835146
Enzinger FM, Shiraki M: Extraskeletal myxoid chondrosarcoma. An analysis of 34 cases. Hum Pathol 3 (3): 421-35, 1972.4261659
McGrory JE, Rock MG, Nascimento AG, et al.: Extraskeletal myxoid chondrosarcoma. Clin Orthop Relat Res (382): 185-90, 2001.11153986
Drilon AD, Popat S, Bhuchar G, et al.: Extraskeletal myxoid chondrosarcoma: a retrospective review from 2 referral centers emphasizing long-term outcomes with surgery and chemotherapy. Cancer 113 (12): 3364-71, 2008.18951519
Hisaoka M, Ishida T, Imamura T, et al.: TFG is a novel fusion partner of NOR1 in extraskeletal myxoid chondrosarcoma. Genes Chromosomes Cancer 40 (4): 325-8, 2004.15188455
Stacchiotti S, Pantaleo MA, Astolfi A, et al.: Activity of sunitinib in extraskeletal myxoid chondrosarcoma. Eur J Cancer 50 (9): 1657-64, 2014.24703573
Leavey PJ, Laack NN, Krailo MD, et al.: Phase III Trial Adding Vincristine-Topotecan-Cyclophosphamide to the Initial Treatment of Patients With Nonmetastatic Ewing Sarcoma: A Children's Oncology Group Report. J Clin Oncol 39 (36): 4029-4038, 2021.34652968
Leuschner I, Radig K, Harms D: Desmoplastic small round cell tumor. Semin Diagn Pathol 13 (3): 204-12, 1996.8875710 97029700
Kushner BH, LaQuaglia MP, Wollner N, et al.: Desmoplastic small round-cell tumor: prolonged progression-free survival with aggressive multimodality therapy. J Clin Oncol 14 (5): 1526-31, 1996.8622067 96208828
Saab R, Khoury JD, Krasin M, et al.: Desmoplastic small round cell tumor in childhood: the St. Jude Children's Research Hospital experience. Pediatr Blood Cancer 49 (3): 274-9, 2007.16685737
Wang LL, Perlman EJ, Vujanic GM, et al.: Desmoplastic small round cell tumor of the kidney in childhood. Am J Surg Pathol 31 (4): 576-84, 2007.17414105
Hayes-Jordan A, LaQuaglia MP, Modak S: Management of desmoplastic small round cell tumor. Semin Pediatr Surg 25 (5): 299-304, 2016.27955733
Arora VC, Price AP, Fleming S, et al.: Characteristic imaging features of desmoplastic small round cell tumour. Pediatr Radiol 43 (1): 93-102, 2013.23179482
Gerald WL, Ladanyi M, de Alava E, et al.: Clinical, pathologic, and molecular spectrum of tumors associated with t(11;22)(p13;q12): desmoplastic small round-cell tumor and its variants. J Clin Oncol 16 (9): 3028-36, 1998.9738572 98408952
Slotkin EK, Bowman AS, Levine MF, et al.: Comprehensive Molecular Profiling of Desmoplastic Small Round Cell Tumor. Mol Cancer Res 19 (7): 1146-1155, 2021.33753552
Chow WA, Yee JK, Tsark W, et al.: Recurrent secondary genomic alterations in desmoplastic small round cell tumors. BMC Med Genet 21 (1): 101, 2020.32393201
Lal DR, Su WT, Wolden SL, et al.: Results of multimodal treatment for desmoplastic small round cell tumors. J Pediatr Surg 40 (1): 251-5, 2005.15868593
Philippe-Chomette P, Kabbara N, Andre N, et al.: Desmoplastic small round cell tumors with EWS-WT1 fusion transcript in children and young adults. Pediatr Blood Cancer 58 (6): 891-7, 2012.22162435
Sedig L, Geiger J, Mody R, et al.: Paratesticular desmoplastic small round cell tumors: A case report and review of the literature. Pediatr Blood Cancer 64 (12): , 2017.28509382
Subbiah V, Lamhamedi-Cherradi SE, Cuglievan B, et al.: Multimodality Treatment of Desmoplastic Small Round Cell Tumor: Chemotherapy and Complete Cytoreductive Surgery Improve Patient Survival. Clin Cancer Res 24 (19): 4865-4873, 2018.29871905
Schwarz RE, Gerald WL, Kushner BH, et al.: Desmoplastic small round cell tumors: prognostic indicators and results of surgical management. Ann Surg Oncol 5 (5): 416-22, 1998 Jul-Aug.9718171 98382297
Goodman KA, Wolden SL, La Quaglia MP, et al.: Whole abdominopelvic radiotherapy for desmoplastic small round-cell tumor. Int J Radiat Oncol Biol Phys 54 (1): 170-6, 2002.12182988 22170814
Osborne EM, Briere TM, Hayes-Jordan A, et al.: Survival and toxicity following sequential multimodality treatment including whole abdominopelvic radiotherapy for patients with desmoplastic small round cell tumor. Radiother Oncol 119 (1): 40-4, 2016.26527430
Atallah V, Honore C, Orbach D, et al.: Role of Adjuvant Radiation Therapy After Surgery for Abdominal Desmoplastic Small Round Cell Tumors. Int J Radiat Oncol Biol Phys 95 (4): 1244-53, 2016.27354131
Hayes-Jordan AA, Coakley BA, Green HL, et al.: Desmoplastic Small Round Cell Tumor Treated with Cytoreductive Surgery and Hyperthermic Intraperitoneal Chemotherapy: Results of a Phase 2 Trial. Ann Surg Oncol 25 (4): 872-877, 2018.29383611
Scalabre A, Philippe-Chomette P, Passot G, et al.: Cytoreductive surgery and hyperthermic intraperitoneal perfusion with chemotherapy in children with peritoneal tumor spread: A French nationwide study over 14 years. Pediatr Blood Cancer 65 (4): , 2018.29286576
Honoré C, Atallah V, Mir O, et al.: Abdominal desmoplastic small round cell tumor without extraperitoneal metastases: Is there a benefit for HIPEC after macroscopically complete cytoreductive surgery? PLoS One 12 (2): e0171639, 2017.28234908
Stiles ZE, Murphy AJ, Anghelescu DL, et al.: Desmoplastic Small Round Cell Tumor: Long-Term Complications After Cytoreduction and Hyperthermic Intraperitoneal Chemotherapy. Ann Surg Oncol 27 (1): 171-178, 2020.30963398
Cook RJ, Wang Z, Arora M, et al.: Clinical outcomes of patients with desmoplastic small round cell tumor of the peritoneum undergoing autologous HCT: a CIBMTR retrospective analysis. Bone Marrow Transplant 47 (11): 1455-8, 2012.22465977
Tarek N, Hayes-Jordan A, Salvador L, et al.: Recurrent desmoplastic small round cell tumor responding to an mTOR inhibitor containing regimen. Pediatr Blood Cancer 65 (1): , 2018.28941151
Kodet R, Newton WA, Sachs N, et al.: Rhabdoid tumors of soft tissues: a clinicopathologic study of 26 cases enrolled on the Intergroup Rhabdomyosarcoma Study. Hum Pathol 22 (7): 674-84, 1991.1712749
Biegel JA, Zhou JY, Rorke LB, et al.: Germ-line and acquired mutations of INI1 in atypical teratoid and rhabdoid tumors. Cancer Res 59 (1): 74-9, 1999.9892189 99107207
Eaton KW, Tooke LS, Wainwright LM, et al.: Spectrum of SMARCB1/INI1 mutations in familial and sporadic rhabdoid tumors. Pediatr Blood Cancer 56 (1): 7-15, 2011.21108436
Lee RS, Stewart C, Carter SL, et al.: A remarkably simple genome underlies highly malignant pediatric rhabdoid cancers. J Clin Invest 122 (8): 2983-8, 2012.22797305
Teplick A, Kowalski M, Biegel JA, et al.: Educational paper: screening in cancer predisposition syndromes: guidelines for the general pediatrician. Eur J Pediatr 170 (3): 285-94, 2011.21210147
Mitchell SG, Pencheva B, Porter CC: Germline Genetics and Childhood Cancer: Emerging Cancer Predisposition Syndromes and Psychosocial Impacts. Curr Oncol Rep 21 (10): 85, 2019.31414239
Foulkes WD, Kamihara J, Evans DGR, et al.: Cancer Surveillance in Gorlin Syndrome and Rhabdoid Tumor Predisposition Syndrome. Clin Cancer Res 23 (12): e62-e67, 2017.28620006
Morgan KM, Siow VS, Strotmeyer S, et al.: Characteristics and Outcomes in Pediatric Non-Central Nervous System Malignant Rhabdoid Tumors: A Report from the National Cancer Database. Ann Surg Oncol 29 (1): 671-678, 2022.34251553
Sultan I, Qaddoumi I, Rodríguez-Galindo C, et al.: Age, stage, and radiotherapy, but not primary tumor site, affects the outcome of patients with malignant rhabdoid tumors. Pediatr Blood Cancer 54 (1): 35-40, 2010.19798737
Nemes K, Bens S, Kachanov D, et al.: Clinical and genetic risk factors define two risk groups of extracranial malignant rhabdoid tumours (eMRT/RTK). Eur J Cancer 142: 112-122, 2021.33249395
Puri DR, Meyers PA, Kraus DH, et al.: Radiotherapy in the multimodal treatment of extrarenal extracranial malignant rhabdoid tumors. Pediatr Blood Cancer 50 (1): 167-9, 2008.16856154
Madigan CE, Armenian SH, Malogolowkin MH, et al.: Extracranial malignant rhabdoid tumors in childhood: the Childrens Hospital Los Angeles experience. Cancer 110 (9): 2061-6, 2007.17828773
Bourdeaut F, Fréneaux P, Thuille B, et al.: Extra-renal non-cerebral rhabdoid tumours. Pediatr Blood Cancer 51 (3): 363-8, 2008.18506766
Wetmore C, Boyett J, Li S, et al.: Alisertib is active as single agent in recurrent atypical teratoid rhabdoid tumors in 4 children. Neuro Oncol 17 (6): 882-8, 2015.25688119
Folpe A, Inwards C, eds.: Bone and Soft Tissue Pathology: A Volume in the Foundations in Diagnostic Pathology. WB Saunders Co, 2010.
Martignoni G, Pea M, Reghellin D, et al.: Molecular pathology of lymphangioleiomyomatosis and other perivascular epithelioid cell tumors. Arch Pathol Lab Med 134 (1): 33-40, 2010.20073603
Bissler JJ, McCormack FX, Young LR, et al.: Sirolimus for angiomyolipoma in tuberous sclerosis complex or lymphangioleiomyomatosis. N Engl J Med 358 (2): 140-51, 2008.18184959
Davies DM, Johnson SR, Tattersfield AE, et al.: Sirolimus therapy in tuberous sclerosis or sporadic lymphangioleiomyomatosis. N Engl J Med 358 (2): 200-3, 2008.18184971
Agaram NP, Sung YS, Zhang L, et al.: Dichotomy of Genetic Abnormalities in PEComas With Therapeutic Implications. Am J Surg Pathol 39 (6): 813-25, 2015.25651471
Armah HB, Parwani AV: Perivascular epithelioid cell tumor. Arch Pathol Lab Med 133 (4): 648-54, 2009.19391667
Alaggio R, Cecchetto G, Martignoni G, et al.: Malignant perivascular epithelioid cell tumor in children: description of a case and review of the literature. J Pediatr Surg 47 (6): e31-40, 2012.22703822
Wagner AJ, Malinowska-Kolodziej I, Morgan JA, et al.: Clinical activity of mTOR inhibition with sirolimus in malignant perivascular epithelioid cell tumors: targeting the pathogenic activation of mTORC1 in tumors. J Clin Oncol 28 (5): 835-40, 2010.20048174
Wagner AJ, Ravi V, Riedel RF, et al.: nab-Sirolimus for Patients With Malignant Perivascular Epithelioid Cell Tumors. J Clin Oncol 39 (33): 3660-3670, 2021.34637337
Laetsch TW, Roy A, Xu L, et al.: Undifferentiated Sarcomas in Children Harbor Clinically Relevant Oncogenic Fusions and Gene Copy-Number Alterations: A Report from the Children's Oncology Group. Clin Cancer Res 24 (16): 3888-3897, 2018.29691299
Randall RL, Albritton KH, Ferney BJ, et al.: Malignant fibrous histiocytoma of soft tissue: an abandoned diagnosis. Am J Orthop 33 (12): 602-8, 2004.15641745
Fletcher CDM, Bridge JA, Hogendoorn P, et al., eds.: WHO Classification of Tumours of Soft Tissue and Bone. 4th ed. IARC Press, 2013.
Alaggio R, Collini P, Randall RL, et al.: Undifferentiated high-grade pleomorphic sarcomas in children: a clinicopathologic study of 10 cases and review of literature. Pediatr Dev Pathol 13 (3): 209-17, 2010 May-Jun.20055602
Daw NC, Billups CA, Pappo AS, et al.: Malignant fibrous histiocytoma and other fibrohistiocytic tumors in pediatric patients: the St. Jude Children's Research Hospital experience. Cancer 97 (11): 2839-47, 2003.12767098
Bjerkehagen B, Smeland S, Walberg L, et al.: Radiation-induced sarcoma: 25-year experience from the Norwegian Radium Hospital. Acta Oncol 47 (8): 1475-82, 2008.18607853
Le Guellec S, Chibon F, Ouali M, et al.: Are peripheral purely undifferentiated pleomorphic sarcomas with MDM2 amplification dedifferentiated liposarcomas? Am J Surg Pathol 38 (3): 293-304, 2014.24525499
Tawbi HA, Burgess M, Bolejack V, et al.: Pembrolizumab in advanced soft-tissue sarcoma and bone sarcoma (SARC028): a multicentre, two-cohort, single-arm, open-label, phase 2 trial. Lancet Oncol 18 (11): 1493-1501, 2017.28988646
Sloan EA, Gupta R, Koelsche C, et al.: Intracranial mesenchymal tumors with FET-CREB fusion are composed of at least two epigenetic subgroups distinct from meningioma and extracranial sarcomas. Brain Pathol 32 (4): e13037, 2022.34821426
Sloan EA, Chiang J, Villanueva-Meyer JE, et al.: Intracranial mesenchymal tumor with FET-CREB fusion-A unifying diagnosis for the spectrum of intracranial myxoid mesenchymal tumors and angiomatoid fibrous histiocytoma-like neoplasms. Brain Pathol 31 (4): e12918, 2021.33141488

## Treatment of Vascular Tumors

Vascular tumors vary from hemangiomas, which are always considered benign, to angiosarcomas, which are highly malignant.[1] Malignant vascular tumors include the following subtypes:

- Epithelioid hemangioendothelioma not otherwise specified (NOS).
- Angiosarcoma.

### Epithelioid Hemangioendothelioma NOS

#### Incidence and outcome

Epithelioid hemangioendothelioma was first described in soft tissue by Weiss and Enzinger in 1982. These tumors can occur in younger patients, but the peak incidence is in the fourth and fifth decades of life. The number of pediatric patients reported in the literature is limited.

Epithelioid hemangioendotheliomas can have an indolent or very aggressive course, with an overall survival rate of 73% at 5 years. There are case reports of patients with untreated multiple lesions who have a very benign course. However, other patients have a very aggressive course. Some pathologists have tried to stratify patients to evaluate risks and adjust treatment, but more research is needed.[2-8]

A multi-institutional case series reported on 24 patients aged 2 to 26 years with epithelioid hemangioendotheliomas.[9][Level of evidence C2] Most patients presented with multiorgan disease. Progression was seen in 63% of patients, with a mean time to progression of 18.4 months (range, 0–72 months).

The presence of effusions, tumor size larger than 3 cm, and a high mitotic index (>3 mitoses/50 high-power fields) have been associated with unfavorable outcomes.[4]

#### Clinical presentation and diagnostic evaluation

Common sites of involvement are liver alone (21%), liver plus lung (18%), lung alone (12%), and bone alone (14%).[4,10,11] Clinical presentation depends on the site of involvement, as follows:

- Liver: Hepatic nodules have central vascularity on ultrasound, contrast-enhancing lesions by computed tomography, and low T1 signal and moderate T2 signal on magnetic resonance imaging. These may be incidental findings in asymptomatic patients, but most patients commonly present with signs or symptoms of cholestasis, including pruritus, jaundice, or scleral icterus.
- Lung: Pulmonary epithelioid hemangioendothelioma may be an asymptomatic finding on chest x-ray or be associated with pleuritic pain, hemoptysis, anemia, and fibrosis.
- Bone: Bone metastasis may be associated with pathological fracture. On x-rays, they are well-defined osteolytic lesions and can be multiple or solitary.
- Soft tissue: Thirty percent of soft tissue cases are associated with metastases. When present, metastatic disease can be very aggressive and have a limited response to chemotherapy.
- Skin: Cutaneous lesions can be raised and nodular or can be warm, red-brown plaques.

#### Genomic alterations and histopathological features

WWTR1::CAMTA1 gene fusions have been found in most patients. Less commonly, YAP1::TFE3 gene fusions have been reported.[2] These gene fusions are not directly targetable with current medications. Monoclonality has been described in multiple liver lesions, suggesting a metastatic process.

Histologically, these lesions are characterized as epithelioid lesions arranged in nests, strands, and trabecular patterns, with infrequent vascular spaces. Features that may be associated with aggressive clinical behavior include cellular atypia, one or more mitoses per 10 high-power fields, an increased proportion of spindled cells, focal necrosis, and metaplastic bone formation.[4]

#### Treatment of epithelioid hemangioendothelioma

Treatment options for epithelioid hemangioendothelioma include the following:

1. Observation.
2. Surgery.
3. Immunotherapy.
4. Targeted therapy.
5. Chemotherapy.
6. Radiation therapy.

For indolent cases, observation is warranted. Surgery is performed when resection is possible. Liver transplant has been used with aggressive liver lesions, both with and without metastases.[4,12-14]

For more aggressive cases, several different drugs have been used, including interferon, thalidomide, sorafenib, pazopanib, and sirolimus.[12,15,16] The most aggressive cases are treated with angiosarcoma-type chemotherapy.

A multi-institutional case series reported on 24 patients aged 2 to 26 years with epithelioid hemangioendothelioma.[9][Level of evidence C2]

- Three patients who were treated with sirolimus had stable disease or partial responses for more than 2.5 years.

A report from 2020 that investigated sirolimus treatment in children aimed to add to the previous experience of sirolimus in adults. A retrospective review identified six pediatric patients with disseminated epithelioid hemangioendothelioma who were treated with sirolimus.[17]

- Four of the six patients demonstrated partial responses or disease stabilization.

A report from the European paediatric Soft Tissue Sarcoma Study Group analyzed ten patients with localized disease and one patient with metastatic disease from two studies.[18] The median age was 14.3 years (range, 9.0–18.8 years). Local therapy was initial primary surgery in seven patients, and five patients received systemic therapy. No patients received radiation therapy.

- After a median follow-up of 50 months (range, 6–176 months), nine patients remained alive and off therapy and two patients died.
- The 5-year progression-free survival rate was 77.1% (95% confidence interval [CI], 34.5%–93.9%).
- The 5-year overall survival rate was 74.1% (95% CI, 28.1%–93.0%).

Patients or families who desire additional disease-directed therapy should consider entering trials of novel therapeutic approaches because no standard agents have demonstrated clinically significant activity.

Regardless of whether a decision is made to pursue disease-directed therapy at the time of progression, palliative care remains a central focus of management. This ensures that quality of life is maximized while attempting to reduce symptoms and stress related to the terminal illness.

#### Treatment options under clinical evaluation for epithelioid hemangioendothelioma

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

##### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Angiosarcoma

#### Incidence and clinical presentation

Angiosarcomas are rare (accounting for 2% of sarcomas), aggressive, vascular tumors that can arise in any part of the body but is more common in soft tissues. Angiosarcoma has an estimated incidence of 2 cases per 1 million people. In the United States, it affects approximately 600 people annually, who are typically aged 60 to 70 years.[19]

Angiosarcomas are extremely rare in children. It is unclear if the pathophysiology of angiosarcomas in children differs from that of angiosarcomas in adults. Cases have been reported in neonates and toddlers, with presentation of multiple cutaneous lesions and liver lesions, some of which are GLUT1 positive.[20-23] Most angiosarcomas involve the skin and superficial soft tissue, although the liver, spleen, and lung can be affected; bone is rarely affected.

Nomenclature of these liver lesions has been difficult and confusing with use of outdated terminology proposed in 1971 (e.g., type I hemangioendothelioma: infantile hemangioma; type II hemangioendothelioma: low-grade angiosarcoma; type III hemangioendothelioma: high-grade angiosarcoma).[21] A report of eight cases of liver angiosarcomas in children highlighted the misuse of the term hemangioendothelioma and the importance of early diagnosis and treatment of these tumors.[24]

#### Risk factors

Established risk factors include the following:[25]

- Vinyl chloride exposure.
- Radiation exposure.
- Chronic lymphedema from any cause, including Stewart-Treves syndrome.

#### Genomic alterations and histopathological features

Angiosarcomas are largely aneuploid tumors. The rare cases of angiosarcoma that arise from benign lesions such as hemangiomas have a distinct pathway that needs to be investigated. MYC amplification is seen in radiation-induced angiosarcoma. KDR variants and FLT4 amplifications have been seen with a frequency of less than 50%.[25]

Histopathological diagnosis can be very difficult because there can be areas of varied atypia. A common feature of angiosarcoma is an irregular network of channels in a dissective pattern along dermal collagen bundles. There is varied cellular shape, size, mitosis, endothelial multilayering, and papillary formation. Epithelioid cells can also be present. Necrosis and hemorrhage are common. Tumors stain for factor VIII, CD31, and CD34. Some liver lesions can mimic infantile hemangiomas and have focal GLUT1 positivity.[21]

#### Treatment of angiosarcoma

Treatment options for angiosarcoma include the following:

1. Surgery (localized disease).
2. Radiation therapy (localized cutaneous disease in adults).
3. Surgery, chemotherapy, and radiation therapy (metastatic disease).
4. Palliative care.

##### Surgery

Localized disease can be cured by aggressive surgery. Complete surgical excision appears to be crucial for the long-term survival of patients with angiosarcomas and lymphangiosarcomas, despite evidence of tumor shrinkage in some patients who were treated with local or systemic therapy.[22,26-28] Data on liver transplant for localized angiosarcomas are limited.[29][Level of evidence C1]

Evidence (surgery):

1. A review of 222 patients (median age, 62 years; range, 15–90 years) reported the following:[28]
  - An overall disease-specific survival (DSS) rate of 38% at 5 years.
  - The 5-year DSS rate was 44% in 138 patients with localized, resected tumors but only 16% in 43 patients with metastases at diagnosis.
2. One case report suggested that liver transplant may contribute to prolonged disease-free survival.[30][Level of evidence C2]

##### Radiation therapy

Localized disease, especially cutaneous angiosarcomas, can be treated with radiation therapy or combined chemotherapy (e.g., paclitaxel) and radiation therapy.[31] Most of these reported cases are in adults.[32] When radiation is used, the doses are high (50–70 Gy), the cutaneous volumes are extensive because of the infiltrating nature of the disease, and regional (draining) nodes are often included, even if clinically negative.[33,34] Because of these factors, radiation therapy is rarely used to treat children.

##### Surgery, chemotherapy, and radiation therapy

Multimodal treatment with surgery, systemic chemotherapy, and radiation therapy is used for metastatic disease, although it is rarely curative.[34,35] Disease control is the objective in patients with metastatic angiosarcomas. Published progression-free survival is between 3 months and 7 months,[36] and the median overall survival (OS) is 14 to 18 months.[37] In both adults and children, the 5-year OS rates are between 20% and 35%.[22,23,38]

One child who was diagnosed with angiosarcoma secondary to malignant transformation from infantile hemangioma responded to treatment with bevacizumab (a monoclonal antibody against vascular endothelial growth factor) combined with systemic chemotherapy.[20,35]

Biologic agents that inhibit angiogenesis have shown activity in adults with angiosarcomas.[21,38]

There is one case report of a pediatric patient with metastatic cardiac angiosarcoma who was successfully treated with conventional chemotherapy, radiation, surgery, and targeted therapies, including pazopanib.[39]

##### Palliative care

Regardless of whether a decision is made to pursue disease-directed therapy at the time of progression, palliative care remains a central focus of management. This ensures that quality of life is maximized while attempting to reduce symptoms and stress related to the terminal illness.

#### Treatment options under clinical evaluation for angiosarcoma

Patients or families who desire additional disease-directed therapy should consider entering trials of novel therapeutic approaches because no standard agents have demonstrated clinically significant activity.

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

##### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Coffin CM, Dehner LP: Vascular tumors in children and adolescents: a clinicopathologic study of 228 tumors in 222 patients. Pathol Annu 28 Pt 1: 97-120, 1993.8416140 93064863
Mehrabi A, Kashfi A, Fonouni H, et al.: Primary malignant hepatic epithelioid hemangioendothelioma: a comprehensive review of the literature with emphasis on the surgical therapy. Cancer 107 (9): 2108-21, 2006.17019735
Haro A, Saitoh G, Tamiya S, et al.: Four-year natural clinical course of pulmonary epithelioid hemangioendothelioma without therapy. Thorac Cancer 6 (4): 544-7, 2015.26273413
Sardaro A, Bardoscia L, Petruzzelli MF, et al.: Epithelioid hemangioendothelioma: an overview and update on a rare vascular tumor. Oncol Rev 8 (2): 259, 2014.25992243
Dong K, Wang XX, Feng JL, et al.: Pathological characteristics of liver biopsies in eight patients with hepatic epithelioid hemangioendothelioma. Int J Clin Exp Pathol 8 (9): 11015-23, 2015.26617819
Adams DM, Hammill A: Other vascular tumors. Semin Pediatr Surg 23 (4): 173-7, 2014.25241094
Xiao Y, Wang C, Song Y, et al.: Primary epithelioid hemangioendothelioma of the kidney: the first case report in a child and literature review. Urology 82 (4): 925-7, 2013.23726166
Reich S, Ringe H, Uhlenberg B, et al.: Epithelioid hemangioendothelioma of the lung presenting with pneumonia and heart rhythm disturbances in a teenage girl. J Pediatr Hematol Oncol 32 (4): 274-6, 2010.20445417
Cournoyer E, Al-Ibraheemi A, Engel E, et al.: Clinical characterization and long-term outcomes in pediatric epithelioid hemangioendothelioma. Pediatr Blood Cancer 67 (2): e28045, 2020.31724797
Daller JA, Bueno J, Gutierrez J, et al.: Hepatic hemangioendothelioma: clinical experience and management strategy. J Pediatr Surg 34 (1): 98-105; discussion 105-6, 1999.10022152 99144750
Ackermann O, Fabre M, Franchi S, et al.: Widening spectrum of liver angiosarcoma in children. J Pediatr Gastroenterol Nutr 53 (6): 615-9, 2011.21832953
Raheja A, Suri A, Singh S, et al.: Multimodality management of a giant skull base hemangioendothelioma of the sphenopetroclival region. J Clin Neurosci 22 (9): 1495-8, 2015.25986183
Ahmad N, Adams DM, Wang J, et al.: Hepatic epithelioid hemangioendothelioma in a patient with hemochromatosis. J Natl Compr Canc Netw 12 (9): 1203-7, 2014.25190690
Otte JB, Zimmerman A: The role of liver transplantation for pediatric epithelioid hemangioendothelioma. Pediatr Transplant 14 (3): 295-7, 2010.20331517
Stacchiotti S, Provenzano S, Dagrada G, et al.: Sirolimus in Advanced Epithelioid Hemangioendothelioma: A Retrospective Case-Series Analysis from the Italian Rare Cancer Network Database. Ann Surg Oncol 23 (9): 2735-44, 2016.27334221
Semenisty V, Naroditsky I, Keidar Z, et al.: Pazopanib for metastatic pulmonary epithelioid hemangioendothelioma-a suitable treatment option: case report and review of anti-angiogenic treatment options. BMC Cancer 15: 402, 2015.25967676
Engel ER, Cournoyer E, Adams DM, et al.: A Retrospective Review of the Use of Sirolimus for Pediatric Patients With Epithelioid Hemangioendothelioma. J Pediatr Hematol Oncol 42 (8): e826-e829, 2020.31714437
Orbach D, Van Noesel MM, Brennan B, et al.: Epithelioid hemangioendothelioma in children: The European Pediatric Soft Tissue Sarcoma Study Group experience. Pediatr Blood Cancer 69 (10): e29882, 2022.35841307
Cioffi A, Reichert S, Antonescu CR, et al.: Angiosarcomas and other sarcomas of endothelial origin. Hematol Oncol Clin North Am 27 (5): 975-88, 2013.24093171
Jeng MR, Fuh B, Blatt J, et al.: Malignant transformation of infantile hemangioma to angiosarcoma: response to chemotherapy with bevacizumab. Pediatr Blood Cancer 61 (11): 2115-7, 2014.24740626
Dehner LP, Ishak KG: Vascular tumors of the liver in infants and children. A study of 30 cases and review of the literature. Arch Pathol 92 (2): 101-11, 1971.5559952
Ferrari A, Casanova M, Bisogno G, et al.: Malignant vascular tumors in children and adolescents: a report from the Italian and German Soft Tissue Sarcoma Cooperative Group. Med Pediatr Oncol 39 (2): 109-14, 2002.12116058 22110969
Deyrup AT, Miettinen M, North PE, et al.: Pediatric cutaneous angiosarcomas: a clinicopathologic study of 10 cases. Am J Surg Pathol 35 (1): 70-5, 2011.21164289
Grassia KL, Peterman CM, Iacobas I, et al.: Clinical case series of pediatric hepatic angiosarcoma. Pediatr Blood Cancer 64 (11): , 2017.28521077
Elliott P, Kleinschmidt I: Angiosarcoma of the liver in Great Britain in proximity to vinyl chloride sites. Occup Environ Med 54 (1): 14-8, 1997.9072028
Lezama-del Valle P, Gerald WL, Tsai J, et al.: Malignant vascular tumors in young patients. Cancer 83 (8): 1634-9, 1998.9781959 98453220
Fata F, O'Reilly E, Ilson D, et al.: Paclitaxel in the treatment of patients with angiosarcoma of the scalp or face. Cancer 86 (10): 2034-7, 1999.10570428 20040119
Lahat G, Dhuka AR, Hallevi H, et al.: Angiosarcoma: clinical and molecular insights. Ann Surg 251 (6): 1098-106, 2010.20485141
Orlando G, Adam R, Mirza D, et al.: Hepatic hemangiosarcoma: an absolute contraindication to liver transplantation--the European Liver Transplant Registry experience. Transplantation 95 (6): 872-7, 2013.23354302
Aldén J, Baecklund F, Psaros Einberg A, et al.: Is primary hepatic angiosarcoma in children an indication for liver transplantation?-A single-centre experience and review of the literature. Pediatr Transplant 25 (8): e14095, 2021.34288297
Roy A, Gabani P, Davis EJ, et al.: Concurrent paclitaxel and radiation therapy for the treatment of cutaneous angiosarcoma. Clin Transl Radiat Oncol 27: 114-120, 2021.33604458
Sanada T, Nakayama H, Irisawa R, et al.: Clinical outcome and dose volume evaluation in patients who undergo brachytherapy for angiosarcoma of the scalp and face. Mol Clin Oncol 6 (3): 334-340, 2017.28451409
Guadagnolo BA, Zagars GK, Araujo D, et al.: Outcomes after definitive treatment for cutaneous angiosarcoma of the face and scalp. Head Neck 33 (5): 661-7, 2011.20960566
Scott MT, Portnow LH, Morris CG, et al.: Radiation therapy for angiosarcoma: the 35-year University of Florida experience. Am J Clin Oncol 36 (2): 174-80, 2013.22314000
Dickson MA, D'Adamo DR, Keohan ML, et al.: Phase II Trial of Gemcitabine and Docetaxel with Bevacizumab in Soft Tissue Sarcoma. Sarcoma 2015: 532478, 2015.26074722
North PE, Waner M, Mizeracki A, et al.: A unique microvascular phenotype shared by juvenile hemangiomas and human placenta. Arch Dermatol 137 (5): 559-70, 2001.11346333
Boye E, Yu Y, Paranya G, et al.: Clonality and altered behavior of endothelial cells from hemangiomas. J Clin Invest 107 (6): 745-52, 2001.11254674
Ravi V, Patel S: Vascular sarcomas. Curr Oncol Rep 15 (4): 347-55, 2013.23852636
Koo J, Knight-Perry J, Galambos C, et al.: Pediatric Metastatic Cardiac Angiosarcoma Successfully Treated With Multimodal Therapy: Case Report and Review of Literature. J Pediatr Hematol Oncol 43 (2): e203-e206, 2021.31725539

## Treatment of Metastatic Childhood Soft Tissue Sarcoma

Standard treatment options for metastatic childhood soft tissue sarcoma include the following:

1. Multimodality therapy using chemotherapy, radiation therapy, and surgical resection of pulmonary metastases.

For treatment options, see the individual tumor type sections of the summary.

The prognosis for children with metastatic soft tissue sarcomas is poor.[1-6] In a prospective randomized trial, chemotherapy with vincristine, dactinomycin, doxorubicin, and cyclophosphamide, with or without dacarbazine, led to tumor responses in one-third of patients with unresectable or metastatic disease. However, the estimated 4-year survival rate was poor. Less than one-third of children survived.[6-8]

Targeted (stereotactic body) radiation therapy is an option for sites of metastasis, particularly the lung.[9] Targeted radiation therapy is also an option for local control or sites of metastasis, including the lungs, bones, and brain,[10,11] particularly in patients for whom the morbidity of resection is a concern or whose life expectancy is limited.[9]

In a prospective trial of children with metastatic soft tissue sarcoma, patients were randomly assigned to receive multiagent chemotherapy with or without the addition of bevacizumab.[12] There was no difference in event-free survival or overall survival between the two study arms.

### Pulmonary Metastases

Generally, a surgical procedure, with resection of all gross disease, should be considered for children with isolated pulmonary metastases.[13] For patients with multiple or recurrent pulmonary metastases, additional surgical procedures can be performed if the morbidity is deemed acceptable. In a retrospective review, patients with synovial sarcoma and pulmonary metastases who underwent complete resection of all metastatic lung lesions had better survival than patients who did not undergo complete resections.[13][Level of evidence C1] Formal segmentectomy, lobectomy, and mediastinal lymph node dissection are unnecessary.[14]

An alternative approach is focused radiation therapy (fractionated stereotactic radiation therapy), which has been successfully used in adults to control lesions. The estimated 5-year survival rate after thoracotomy for pulmonary metastasectomy has ranged from 10% to 58% in adult studies.[9]

### References

Demetri GD, Elias AD: Results of single-agent and combination chemotherapy for advanced soft tissue sarcomas. Implications for decision making in the clinic. Hematol Oncol Clin North Am 9 (4): 765-85, 1995.7490240 96015093
Elias A, Ryan L, Sulkes A, et al.: Response to mesna, doxorubicin, ifosfamide, and dacarbazine in 108 patients with metastatic or unresectable sarcoma and no prior chemotherapy. J Clin Oncol 7 (9): 1208-16, 1989.2504890 89361554
Edmonson JH, Ryan LM, Blum RH, et al.: Randomized comparison of doxorubicin alone versus ifosfamide plus doxorubicin or mitomycin, doxorubicin, and cisplatin against advanced soft tissue sarcomas. J Clin Oncol 11 (7): 1269-75, 1993.8315424 93301660
Rao BN: Nonrhabdomyosarcoma in children: prognostic factors influencing survival. Semin Surg Oncol 9 (6): 524-31, 1993 Nov-Dec.8284572 94112439
deCou JM, Rao BN, Parham DM, et al.: Malignant peripheral nerve sheath tumors: the St. Jude Children's Research Hospital experience. Ann Surg Oncol 2 (6): 524-9, 1995.8591083 96126398
Pappo AS, Rao BN, Jenkins JJ, et al.: Metastatic nonrhabdomyosarcomatous soft-tissue sarcomas in children and adolescents: the St. Jude Children's Research Hospital experience. Med Pediatr Oncol 33 (2): 76-82, 1999.10398180 99326940
Pratt CB, Pappo AS, Gieser P, et al.: Role of adjuvant chemotherapy in the treatment of surgically resected pediatric nonrhabdomyosarcomatous soft tissue sarcomas: A Pediatric Oncology Group Study. J Clin Oncol 17 (4): 1219, 1999.10561182 20029911
Pratt CB, Maurer HM, Gieser P, et al.: Treatment of unresectable or metastatic pediatric soft tissue sarcomas with surgery, irradiation, and chemotherapy: a Pediatric Oncology Group study. Med Pediatr Oncol 30 (4): 201-9, 1998.9473754 98134023
Dhakal S, Corbin KS, Milano MT, et al.: Stereotactic body radiotherapy for pulmonary metastases from soft-tissue sarcomas: excellent local lesion control and improved patient survival. Int J Radiat Oncol Biol Phys 82 (2): 940-5, 2012.21277105
Howard TP, Boyle PJ, Marcus KJ, et al.: Clinical outcomes for pediatric patients receiving radiotherapy for solid tumor central nervous system metastases. Pediatr Blood Cancer 68 (12): e29331, 2021.34569132
Cameron AL, Elze MC, Casanova M, et al.: The Impact of Radiation Therapy in Children and Adolescents With Metastatic Rhabdomyosarcoma. Int J Radiat Oncol Biol Phys 111 (4): 968-978, 2021.34217789
Ferrari A, Merks JHM, Chisholm JC, et al.: Outcomes of metastatic non-rhabdomyosarcoma soft tissue sarcomas (NRSTS) treated within the BERNIE study: a randomised, phase II study evaluating the addition of bevacizumab to chemotherapy. Eur J Cancer 130: 72-80, 2020.32179448
Stanelle EJ, Christison-Lagay ER, Wolden SL, et al.: Pulmonary metastasectomy in pediatric/adolescent patients with synovial sarcoma: an institutional review. J Pediatr Surg 48 (4): 757-63, 2013.23583130
Putnam JB, Roth JA: Surgical treatment for pulmonary metastases from sarcoma. Hematol Oncol Clin North Am 9 (4): 869-87, 1995.7490246 96015099

## Treatment of Progressive or Recurrent Childhood Soft Tissue Sarcoma

With the possible exception of infants with infantile fibrosarcoma, the prognosis for patients with progressive or recurrent disease is poor. No prospective trial has demonstrated that enhanced local control of pediatric soft tissue sarcomas will ultimately improve survival. Therefore, treatment should be individualized for the site of recurrence, biological characteristics of the tumor (e.g., grade, invasiveness, and size), previous therapies, and individual patient considerations. All patients with recurrent tumors should consider participating in clinical trials.

Published results of two studies addressed the outcomes of children with relapsed synovial sarcoma. Most patients in one study had distant relapse (29 of 44 patients),[1] while most patients in the second study had local relapse (27 of 37 patients).[2] Distant recurrence was a poor prognostic variable, while tumor resectability at relapse (as manifested by extremity recurrence) was associated with a better outcome in both studies.

Resection is the standard treatment for recurrent pediatric nonrhabdomyosarcomatous soft tissue sarcomas. If the patient has not yet received radiation therapy, postoperative radiation should be considered after local excision of the recurrent tumor. Limb-sparing procedures with postoperative brachytherapy have been evaluated in adults but have not been studied extensively in children. For some children with extremity sarcomas who have received previous radiation therapy, amputation may be the only therapeutic option.

Treatment options for progressive or recurrent disease include the following:

1. Surgery.
2. Chemotherapy.
3. Tyrosine kinase inhibitors.
4. Immune checkpoint inhibitors.

### Surgery

Evidence (surgery):

1. Surgical excision of local recurrence.
  a. An Italian review of 73 patients with recurrent malignant peripheral nerve sheath tumors found that most relapses were local.[3][Level of evidence C1]
    - Multivariate analysis showed that the factors associated with improved survival were no tumor invasiveness at initial diagnosis (stage T1), time of recurrence more than 12 months after initial diagnosis, and achievement of a second complete response with surgical removal of the recurrence(s).
    - Only 15.8% of patients who had complete surgical excisions of local recurrence(s) were alive at 5 years.
2. Surgical excision of isolated pulmonary occurrence.
  a. Pulmonary metastasectomy may achieve prolonged disease control for some patients.[4]
    - A large, retrospective analysis showed that patients with recurrent soft tissue sarcoma and isolated local relapse had a better prognosis and resection of pulmonary metastases improved the probability of survival.[5]
    - In 31 children and adolescents younger than 23 years with pulmonary metastases from synovial sarcoma, complete resection of lung metastases appeared to prolong survival when compared with ten other patients who were not candidates for metastasectomy.[6][Level of evidence C1]
3. Surgical excision of local recurrence followed by radiation therapy or brachytherapy (if no previous radiation therapy was given).
4. Limb amputation (only for some children with extremity sarcomas that have already received radiation therapy).

### Chemotherapy

Chemotherapy agents that have been used to treat recurrent soft tissue sarcomas include the following:

- Gemcitabine and docetaxel.[7]
- Trabectedin.[8-10]

### Tyrosine Kinase Inhibitors

Evidence (tyrosine kinase inhibitors):

1. Pazopanib. The U.S. Food and Drug Administration approved pazopanib for use in patients with recurrent soft tissue sarcoma. The clinical trial that led to the approval was limited to adults. The study demonstrated disease stabilization and prolonged time to progression; it did not demonstrate improved overall survival.[11]
  - A phase I trial of pazopanib reported one partial response in a patient with desmoplastic small round cell tumor and prolonged disease stabilization in eight patients with recurrent sarcomas.[12][Level of evidence B4]
  - One 13-year-old boy and one 14-year-old girl with multiply recurrent synovial sarcoma and lung metastases had responses to pazopanib for 14 and 15 months, respectively.[13][Level of evidence C2]

### Immune Checkpoint Inhibitors

Evidence (immune checkpoint inhibitors):

1. Pembrolizumab. The Sarcoma Alliance for Research through Collaboration conducted a phase II trial of the checkpoint inhibitor pembrolizumab in patients aged 18 years and older with recurrent soft tissue sarcoma.[14][Level of evidence C3]
  - Seven of 40 patients (18%) with soft tissue sarcoma had objective responses.
  - Four of ten patients (40%) with undifferentiated pleomorphic sarcoma, two of ten patients (20%) with liposarcoma, and one of ten patients (10%) with synovial sarcoma had objective responses.
  - No patients with leiomyosarcoma (n = 10) had an objective response.

### Treatment Options Under Clinical Evaluation

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Ferrari A, De Salvo GL, Dall'Igna P, et al.: Salvage rates and prognostic factors after relapse in children and adolescents with initially localised synovial sarcoma. Eur J Cancer 48 (18): 3448-55, 2012.22835783
Soole F, Maupain C, Defachelles AS, et al.: Synovial sarcoma relapses in children and adolescents: prognostic factors, treatment, and outcome. Pediatr Blood Cancer 61 (8): 1387-93, 2014.24664883
Bergamaschi L, Bisogno G, Manzitti C, et al.: Salvage rates and prognostic factors after relapse in children and adolescents with malignant peripheral nerve sheath tumors. Pediatr Blood Cancer 65 (2): , 2018.28926683
Belal A, Salah E, Hajjar W, et al.: Pulmonary metastatectomy for soft tissue sarcomas: is it valuable? J Cardiovasc Surg (Torino) 42 (6): 835-40, 2001.11698958 21555143
Zagars GK, Ballo MT, Pisters PW, et al.: Prognostic factors for disease-specific survival after first relapse of soft-tissue sarcoma: analysis of 402 patients with disease relapse after initial conservative surgery and radiotherapy. Int J Radiat Oncol Biol Phys 57 (3): 739-47, 2003.14529779
Stanelle EJ, Christison-Lagay ER, Wolden SL, et al.: Pulmonary metastasectomy in pediatric/adolescent patients with synovial sarcoma: an institutional review. J Pediatr Surg 48 (4): 757-63, 2013.23583130
Maki RG, Wathen JK, Patel SR, et al.: Randomized phase II study of gemcitabine and docetaxel compared with gemcitabine alone in patients with metastatic soft tissue sarcomas: results of sarcoma alliance for research through collaboration study 002 [corrected]. J Clin Oncol 25 (19): 2755-63, 2007.17602081
Le Cesne A, Cresta S, Maki RG, et al.: A retrospective analysis of antitumour activity with trabectedin in translocation-related sarcomas. Eur J Cancer 48 (16): 3036-44, 2012.22749255
Garcia-Carbonero R, Supko JG, Maki RG, et al.: Ecteinascidin-743 (ET-743) for chemotherapy-naive patients with advanced soft tissue sarcomas: multicenter phase II and pharmacokinetic study. J Clin Oncol 23 (24): 5484-92, 2005.16110008
Garcia-Carbonero R, Supko JG, Manola J, et al.: Phase II and pharmacokinetic study of ecteinascidin 743 in patients with progressive sarcomas of soft tissues refractory to chemotherapy. J Clin Oncol 22 (8): 1480-90, 2004.15084621
van der Graaf WT, Blay JY, Chawla SP, et al.: Pazopanib for metastatic soft-tissue sarcoma (PALETTE): a randomised, double-blind, placebo-controlled phase 3 trial. Lancet 379 (9829): 1879-86, 2012.22595799
Glade Bender JL, Lee A, Reid JM, et al.: Phase I pharmacokinetic and pharmacodynamic study of pazopanib in children with soft tissue sarcoma and other refractory solid tumors: a children's oncology group phase I consortium report. J Clin Oncol 31 (24): 3034-43, 2013.23857966
Casanova M, Basso E, Magni C, et al.: Response to pazopanib in two pediatric patients with pretreated relapsing synovial sarcoma. Tumori 103 (1): e1-e3, 2017.27647230
Tawbi HA, Burgess M, Bolejack V, et al.: Pembrolizumab in advanced soft-tissue sarcoma and bone sarcoma (SARC028): a multicentre, two-cohort, single-arm, open-label, phase 2 trial. Lancet Oncol 18 (11): 1493-1501, 2017.28988646

## Latest Updates to This Summary (04/21/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

General Information About Childhood Soft Tissue Sarcoma

Revised Table 2 to include ROS1 as a gene involved in inflammatory myofibroblastic tumor (cited Mariño-Enríquez et al. and Lovly et al. as references 70 and 71, respectively).

Treatment Option Overview for Childhood Soft Tissue Sarcoma

Revised text to state that in the Children's Oncology Group (COG) ARST0332 study, if the central review surgeon deemed the tumor unresectable without loss of limb, form, or function, the patient was treated in arm C with neoadjuvant radiation therapy. Surgery was performed 4 to 6 weeks after the completion of radiation therapy. This early surgery allowed for decreased morbidity, better wound healing, and more complete surgical resection. Also revised text to state that while there should be an emphasis on achieving negative margins without loss of form or function, given the variability of chemosensitivity of such diverse tumors, it may be better to tailor the resection to histology for each patient.

Treatment of Fibroblastic and Myofibroblastic Tumors

Added text about the results of a COG trial of larotrectinib in 33 children with NTRK fusion–positive solid tumors, including 18 patients with infantile fibrosarcoma (cited Laetsch et al. as reference 100).

Added text to state that a study by the Ultra-Rare Sarcoma Working Group examined 32 patients with low-grade fibromyxoid sarcoma and rare occurrences of distant metastases. Most metastases occurred in the lungs. Treatments varied, and minimal responses were observed to anthracycline-based and gemcitabine-based regimens with trabectidin. However, there were few patients in each treatment group (cited Giani et al. as reference 111).

Treatment of Tumors of Uncertain Differentiation

Added text about the results of an open-label, international, phase II study that enrolled patients with previously treated metastatic or unresectable synovial sarcoma and myxoid round cell liposarcoma. Fifty-two patients with HLA-A*02 and tumors that expressed melanoma-associated antigen A4 (MAGE-A4) received a single intravenous dose of afamitresgene autoleucel (afami-cel) after lymphodepletion (cited D'Angelo et al. as reference 53). Also added text to state that the data from this trial led to U.S. Food and Drug Administration approval of afami-cel in adults with unresectable or metastatic synovial sarcoma who have received prior chemotherapy, are HLA-A*02 positive, and whose tumors express the MAGE-A4 antigen.

Added atezolizumab as a targeted therapy that has been studied in patients with advanced alveolar soft part sarcoma. Also added text about the results of a phase II trial of 52 patients older than 2 years who were treated with atezolizumab (cited Chen et al. as reference 82).

Added Intracranial Mesenchymal Tumor as a new subsection.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of childhood soft tissue sarcoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Soft Tissue Sarcoma Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Louis S. Constine, MD (James P. Wilmot Cancer Center at University of Rochester Medical Center)
- Holcombe Edwin Grier, MD
- Andrea A. Hayes-Dixon, MD, FACS, FAAP (Howard University)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Malcolm A. Smith, MD, PhD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Soft Tissue Sarcoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/soft-tissue-sarcoma/hp/child-soft-tissue-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389361]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).